# BRCA1 and BRCA2: Cancer Risks and Management (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about BRCA1/BRCA2 (hereditary breast and ovarian cancer) cancer risks and management. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines for recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Genetics

Germline pathogenic variants in BRCA1/BRCA2 are associated with ovarian cancer, fallopian tube cancer, primary peritoneal cancer, male breast cancer, prostate cancer, pancreatic cancer, and early-onset breast cancer. BRCA1/BRCA2-associated cancer risks are inherited in an autosomal dominant manner.

### Prevalence of BRCA1/2 Pathogenic Variants

Several studies have assessed the frequency of BRCA1 or BRCA2 pathogenic variants in women with breast or ovarian cancers.[1,2] Approximately 1 in 400 to 1 in 800 individuals in the general population (excluding those with Ashkenazi Jewish [AJ] ancestry) may carry a germline pathogenic variant in BRCA1 or BRCA2.[3-5]

Among the general population, the likelihood of having any BRCA pathogenic variant is as follows:

- Women with breast cancer (at any age): 1 in 50 (2%).[6]
- Women with breast cancer (younger than age 40 y): 1 in 10 (10%).[2,7,8]
- Men with breast cancer (at any age): 1 in 20 (5%).[9]
- Women with ovarian cancer (at any age): 1 in 8 to 1 in 10 (10%–15%).[10-12]

BRCA1/2 pathogenic variants are not currently associated with genetic anticipation, despite suggestive findings from a few studies.[13- 15]

#### BRCA1/2 founder pathogenic variants

The same pathogenic variant can be found in multiple unrelated families due to the founder effect (a pathogenic variant identified in a contemporary population that can be traced to a small group of founders isolated by geographic, cultural, or other factors). The presence of these founder pathogenic variants have practical implications for genetic testing.

Founder pathogenic variants have been observed in multiple population groups. In individuals with AJ ancestry, two specific BRCA1 pathogenic variants (185delAG and 5382insC) and one BRCA2 pathogenic variant (6174delT) are common. However, nonfounder BRCA pathogenic variants have also been reported at a rate of 3% to 15% in the AJ population.[16-18]

Among AJ individuals, the likelihood of having a BRCA pathogenic variant is as follows:

- General AJ population: 1 in 40 (1.1%–2.5%).[19-21]
- Women with breast cancer (at any age): 1 in 10 (10%).[22]
- Women with breast cancer (younger than age 40 y): 1 in 3 (30%–35%).[22-24]
- Men with breast cancer (at any age): 1 in 5 (19%).[25]
- Women with ovarian cancer or primary peritoneal cancer (at any age): 1 in 3 (36%–41%).[26-28]

Some laboratories offer testing for ethnic-specific variants (particularly the three AJ founder variants). However, searching only for the AJ founder variants increases the risk of receiving a false-negative genetic test result (i.e., missing a nonfounder BRCA1/2 pathogenic variant or a pathogenic variant in another cancer susceptibility gene).[16-18]

Founder pathogenic variants have been observed in other non-AJ racial and ethnic groups, such as groups of Icelandic, Hispanic, West African, French Canadian, Polish, Sephardic Jewish, and Bahamian descent.[29-36]

#### BRCA1/2 de novo pathogenic variant rate

The spontaneous pathogenic variant rate (de novo pathogenic variant rate) in the BRCA genes is thought to be 5% or less, based on data from limited studies.[37-45] However, these estimates of spontaneous pathogenic variant rates in the BRCA genes seem to overlap with the estimates of nonpaternity rates in various populations (0.6%–3.3%),[46-48] making the de novo pathogenic variant rate for these genes relatively low.

### Detection of BRCA1/2 Variants

Variant-screening methods have differing sensitivities. Large genomic alterations such as translocations, inversions, deletions, or insertions are missed by most variant-screening techniques, including direct DNA sequencing. However, testing for these alterations is commercially available. Such rearrangements may be responsible for 12% to 18% of BRCA1 inactivating variants but are seen less frequently in the BRCA2 gene and in individuals of AJ descent.[49-55] Furthermore, studies have suggested that these rearrangements may be seen more frequently in Hispanic and Caribbean populations.[30,53,55]

### Indications for BRCA1/2 Genetic Testing

Several professional organizations and expert panels, including the American Society of Clinical Oncology,[56] the National Comprehensive Cancer Network,[57] the American Society of Human Genetics,[58] the American College of Medical Genetics and Genomics,[59] the National Society of Genetic Counselors,[59] the U.S. Preventive Services Task Force,[60] and the Society of Gynecologic Oncologists,[61] have developed clinical criteria and practice guidelines that can help health care providers identify individuals who may have a BRCA1 or BRCA2 pathogenic variant. For more information, see the Indications for hereditary breast and gynecologic cancers genetic testing section in Genetics of Breast and Gynecologic Cancers. For more information about models that can be used to estimate an individual's chance of carrying a BRCA1 or BRCA2 pathogenic variant, see the Models for Predicting the Likelihood of a BRCA1/BRCA2 Pathogenic Variant section in Genetics of Breast and Gynecologic Cancers.

### Related Conditions

Fanconi anemia, a rare inherited condition, may be associated with biallelic pathogenic variants in some breast cancer susceptibility genes, including BRCA2. For more information, see the Fanconi anemia genes section in Genetics of Breast and Gynecologic Cancers.

### References

John EM, Miron A, Gong G, et al.: Prevalence of pathogenic BRCA1 mutation carriers in 5 US racial/ethnic groups. JAMA 298 (24): 2869-76, 2007.18159056
Malone KE, Daling JR, Doody DR, et al.: Prevalence and predictors of BRCA1 and BRCA2 mutations in a population-based study of breast cancer in white and black American women ages 35 to 64 years. Cancer Res 66 (16): 8297-308, 2006.16912212
Ford D, Easton DF, Peto J: Estimates of the gene frequency of BRCA1 and its contribution to breast and ovarian cancer incidence. Am J Hum Genet 57 (6): 1457-62, 1995.8533776
Whittemore AS, Gong G, John EM, et al.: Prevalence of BRCA1 mutation carriers among U.S. non-Hispanic Whites. Cancer Epidemiol Biomarkers Prev 13 (12): 2078-83, 2004.15598764
Prevalence and penetrance of BRCA1 and BRCA2 mutations in a population-based series of breast cancer cases. Anglian Breast Cancer Study Group. Br J Cancer 83 (10): 1301-8, 2000.11044354
Papelard H, de Bock GH, van Eijk R, et al.: Prevalence of BRCA1 in a hospital-based population of Dutch breast cancer patients. Br J Cancer 83 (6): 719-24, 2000.10952774 20411117
Loman N, Johannsson O, Kristoffersson U, et al.: Family history of breast and ovarian cancers and BRCA1 and BRCA2 mutations in a population-based series of early-onset breast cancer. J Natl Cancer Inst 93 (16): 1215-23, 2001.11504767 21396264
Newman B, Mu H, Butler LM, et al.: Frequency of breast cancer attributable to BRCA1 in a population-based series of American women. JAMA 279 (12): 915-21, 1998.9544765 98204325
Basham VM, Lipscombe JM, Ward JM, et al.: BRCA1 and BRCA2 mutations in a population-based study of male breast cancer. Breast Cancer Res 4 (1): R2, 2002.11879560 21869043
Risch HA, McLaughlin JR, Cole DE, et al.: Prevalence and penetrance of germline BRCA1 and BRCA2 mutations in a population series of 649 women with ovarian cancer. Am J Hum Genet 68 (3): 700-10, 2001.11179017 21090540
Rubin SC, Blackwood MA, Bandera C, et al.: BRCA1, BRCA2, and hereditary nonpolyposis colorectal cancer gene mutations in an unselected ovarian cancer population: relationship to family history and implications for genetic testing. Am J Obstet Gynecol 178 (4): 670-7, 1998.9579428 98239031
Pal T, Permuth-Wey J, Betts JA, et al.: BRCA1 and BRCA2 mutations account for a large proportion of ovarian carcinoma cases. Cancer 104 (12): 2807-16, 2005.16284991
Guindalini RS, Song A, Fackenthal JD, et al.: Genetic anticipation in BRCA1/BRCA2 families after controlling for ascertainment bias and cohort effect. Cancer 122 (12): 1913-20, 2016.26992017
Agranat S, Baris H, Kedar I, et al.: Earlier Age of Breast Cancer Onset in Israeli BRCA Carriers-Is it a Real Phenomenon? Breast J 22 (6): 662-666, 2016.27533489
Litton JK, Ready K, Chen H, et al.: Earlier age of onset of BRCA mutation-related cancers in subsequent generations. Cancer 118 (2): 321-5, 2012.21913181
Frank TS, Deffenbaugh AM, Reid JE, et al.: Clinical characteristics of individuals with germline mutations in BRCA1 and BRCA2: analysis of 10,000 individuals. J Clin Oncol 20 (6): 1480-90, 2002.11896095 21893312
Rosenthal E, Moyes K, Arnell C, et al.: Incidence of BRCA1 and BRCA2 non-founder mutations in patients of Ashkenazi Jewish ancestry. Breast Cancer Res Treat 149 (1): 223-7, 2015.25476495
Frey MK, Kopparam RV, Ni Zhou Z, et al.: Prevalence of nonfounder BRCA1/2 mutations in Ashkenazi Jewish patients presenting for genetic testing at a hereditary breast and ovarian cancer center. Cancer 125 (5): 690-697, 2019.30480775
Struewing JP, Hartge P, Wacholder S, et al.: The risk of cancer associated with specific mutations of BRCA1 and BRCA2 among Ashkenazi Jews. N Engl J Med 336 (20): 1401-8, 1997.9145676 97274028
Gabai-Kapara E, Lahad A, Kaufman B, et al.: Population-based screening for breast and ovarian cancer risk due to BRCA1 and BRCA2. Proc Natl Acad Sci U S A 111 (39): 14205-10, 2014.25192939
Metcalfe KA, Poll A, Royer R, et al.: Screening for founder mutations in BRCA1 and BRCA2 in unselected Jewish women. J Clin Oncol 28 (3): 387-91, 2010.20008623
King MC, Marks JH, Mandell JB, et al.: Breast and ovarian cancer risks due to inherited mutations in BRCA1 and BRCA2. Science 302 (5645): 643-6, 2003.14576434 22938359
Gershoni-Baruch R, Dagan E, Fried G, et al.: Significantly lower rates of BRCA1/BRCA2 founder mutations in Ashkenazi women with sporadic compared with familial early onset breast cancer. Eur J Cancer 36 (8): 983-6, 2000.10885601 20340110
Hodgson SV, Heap E, Cameron J, et al.: Risk factors for detecting germline BRCA1 and BRCA2 founder mutations in Ashkenazi Jewish women with breast or ovarian cancer. J Med Genet 36 (5): 369-73, 1999.10353781 99280248
Struewing JP, Coriaty ZM, Ron E, et al.: Founder BRCA1/2 mutations among male patients with breast cancer in Israel. Am J Hum Genet 65 (6): 1800-2, 1999.10577940 20046921
Hirsh-Yechezkel G, Chetrit A, Lubin F, et al.: Population attributes affecting the prevalence of BRCA mutation carriers in epithelial ovarian cancer cases in Israel. Gynecol Oncol 89 (3): 494-8, 2003.12798717 22683315
Moslehi R, Chu W, Karlan B, et al.: BRCA1 and BRCA2 mutation analysis of 208 Ashkenazi Jewish women with ovarian cancer. Am J Hum Genet 66 (4): 1259-72, 2000.10739756
Levine DA, Argenta PA, Yee CJ, et al.: Fallopian tube and primary peritoneal carcinomas associated with BRCA mutations. J Clin Oncol 21 (22): 4222-7, 2003.14615451
Weitzel JN, Lagos V, Blazer KR, et al.: Prevalence of BRCA mutations and founder effect in high-risk Hispanic families. Cancer Epidemiol Biomarkers Prev 14 (7): 1666-71, 2005.16030099
Weitzel JN, Lagos VI, Herzog JS, et al.: Evidence for common ancestral origin of a recurring BRCA1 genomic rearrangement identified in high-risk Hispanic families. Cancer Epidemiol Biomarkers Prev 16 (8): 1615-20, 2007.17646271
Mefford HC, Baumbach L, Panguluri RC, et al.: Evidence for a BRCA1 founder mutation in families of West African ancestry. Am J Hum Genet 65 (2): 575-8, 1999.10417303
Tonin PN, Mes-Masson AM, Futreal PA, et al.: Founder BRCA1 and BRCA2 mutations in French Canadian breast and ovarian cancer families. Am J Hum Genet 63 (5): 1341-51, 1998.9792861
Gal I, Gershoni Baruch R, Haber D, et al.: The 1100delAT BRCA1 and the 8765delAG BRCA2 mutations: occurrence in high-risk non-Ashkenazi Jews and haplotype comparison of Jewish and non-Jewish carriers. Fam Cancer 3 (1): 11-4, 2004.15131400
Szwiec M, Jakubowska A, Górski B, et al.: Recurrent mutations of BRCA1 and BRCA2 in Poland: an update. Clin Genet 87 (3): 288-92, 2015.24528374
Sagi M, Eilat A, Ben Avi L, et al.: Two BRCA1/2 founder mutations in Jews of Sephardic origin. Fam Cancer 10 (1): 59-63, 2011.21063910
Donenberg T, Lunn J, Curling D, et al.: A high prevalence of BRCA1 mutations among breast cancer patients from the Bahamas. Breast Cancer Res Treat 125 (2): 591-6, 2011.20838878
De Leeneer K, Coene I, Crombez B, et al.: Prevalence of BRCA1/2 mutations in sporadic breast/ovarian cancer patients and identification of a novel de novo BRCA1 mutation in a patient diagnosed with late onset breast and ovarian cancer: implications for genetic testing. Breast Cancer Res Treat 132 (1): 87-95, 2012.21553119
Diez O, Gutiérrez-Enríquez S, Mediano C, et al.: A novel de novo BRCA2 mutation of paternal origin identified in a Spanish woman with early onset bilateral breast cancer. Breast Cancer Res Treat 121 (1): 221-5, 2010.19649703
Garcia-Casado Z, Romero I, Fernandez-Serra A, et al.: A de novo complete BRCA1 gene deletion identified in a Spanish woman with early bilateral breast cancer. BMC Med Genet 12: 134, 2011.21989022
Hansen TV, Bisgaard ML, Jønson L, et al.: Novel de novo BRCA2 mutation in a patient with a family history of breast cancer. BMC Med Genet 9: 58, 2008.18597679
Kwong A, Ng EK, Tang EY, et al.: A novel de novo BRCA1 mutation in a Chinese woman with early onset breast cancer. Fam Cancer 10 (2): 233-7, 2011.21404118
Marshall M, Solomon S, Lawrence Wickerham D: Case report: de novo BRCA2 gene mutation in a 35-year-old woman with breast cancer. Clin Genet 76 (5): 427-30, 2009.19796187
Robson M, Scheuer L, Nafa K, et al.: Unique de novo mutation of BRCA2 in a woman with early onset breast cancer. J Med Genet 39 (2): 126-8, 2002.11836363
Tesoriero A, Andersen C, Southey M, et al.: De novo BRCA1 mutation in a patient with breast cancer and an inherited BRCA2 mutation. Am J Hum Genet 65 (2): 567-9, 1999.10417300
van der Luijt RB, van Zon PH, Jansen RP, et al.: De novo recurrent germline mutation of the BRCA2 gene in a patient with early onset breast cancer. J Med Genet 38 (2): 102-5, 2001.11158174
Anderson KG: How well does paternity confidence match actual paternity? Evidence from worldwide nonpaternity rates. Curr Anthropol 47 (3): 513-20, 2006. Also available online (http://www.jstor.org/stable/10.1086/504167). Last accessed May 24, 2024.
Sasse G, Müller H, Chakraborty R, et al.: Estimating the frequency of nonpaternity in Switzerland. Hum Hered 44 (6): 337-43, 1994 Nov-Dec.7860087
Voracek M, Haubner T, Fisher ML: Recent decline in nonpaternity rates: a cross-temporal meta-analysis. Psychol Rep 103 (3): 799-811, 2008.19320216
Unger MA, Nathanson KL, Calzone K, et al.: Screening for genomic rearrangements in families with breast and ovarian cancer identifies BRCA1 mutations previously missed by conformation-sensitive gel electrophoresis or sequencing. Am J Hum Genet 67 (4): 841-50, 2000.10978226 20442031
Walsh T, Casadei S, Coats KH, et al.: Spectrum of mutations in BRCA1, BRCA2, CHEK2, and TP53 in families at high risk of breast cancer. JAMA 295 (12): 1379-88, 2006.16551709
Palma MD, Domchek SM, Stopfer J, et al.: The relative contribution of point mutations and genomic rearrangements in BRCA1 and BRCA2 in high-risk breast cancer families. Cancer Res 68 (17): 7006-14, 2008.18703817
Stadler ZK, Saloustros E, Hansen NA, et al.: Absence of genomic BRCA1 and BRCA2 rearrangements in Ashkenazi breast and ovarian cancer families. Breast Cancer Res Treat 123 (2): 581-5, 2010.20221693
Judkins T, Rosenthal E, Arnell C, et al.: Clinical significance of large rearrangements in BRCA1 and BRCA2. Cancer 118 (21): 5210-6, 2012.22544547
Shannon KM, Rodgers LH, Chan-Smutko G, et al.: Which individuals undergoing BRACAnalysis need BART testing? Cancer Genet 204 (8): 416-22, 2011.21962891
Jackson SA, Davis AA, Li J, et al.: Characteristics of individuals with breast cancer rearrangements in BRCA1 and BRCA2. Cancer 120 (10): 1557-64, 2014.24522996
Robson ME, Storm CD, Weitzel J, et al.: American Society of Clinical Oncology policy statement update: genetic and genomic testing for cancer susceptibility. J Clin Oncol 28 (5): 893-901, 2010.20065170
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Breast, Ovarian, and Pancreatic. Version 2.2024. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2023. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_bop.pdf) Last accessed September 18, 2024.
Statement of the American Society of Human Genetics on genetic testing for breast and ovarian cancer predisposition. Am J Hum Genet 55 (5): i-iv, 1994.7977337 95067940
Hampel H, Bennett RL, Buchanan A, et al.: A practice guideline from the American College of Medical Genetics and Genomics and the National Society of Genetic Counselors: referral indications for cancer predisposition assessment. Genet Med 17 (1): 70-87, 2015.25394175
Owens DK, Davidson KW, Krist AH, et al.: Risk Assessment, Genetic Counseling, and Genetic Testing for BRCA-Related Cancer: US Preventive Services Task Force Recommendation Statement. JAMA 322 (7): 652-665, 2019.31429903
Lancaster JM, Powell CB, Kauff ND, et al.: Society of Gynecologic Oncologists Education Committee statement on risk assessment for inherited gynecologic cancer predispositions. Gynecol Oncol 107 (2): 159-62, 2007.17950381

## Cancer Risks, Spectrum, and Characteristics

The proportion of individuals who carry a hereditary cancer syndrome pathogenic variant and develop cancer is called penetrance. (Refer to the Penetrance of Inherited Susceptibility to Hereditary Breast and/or Gynecologic Cancers section of Genetics of Breast and Gynecologic Cancers for more information.) While numerous studies have estimated cancer risks in carriers of BRCA1 and BRCA2 pathogenic variants, making precise penetrance estimates in an individual carrier is difficult.

Table 1. Spectrum of Cancers in Carriers of BRCA1 and BRCA2 Pathogenic Variants

Cancer Sites [1-9] | BRCA1 | | BRCA2
| Strength of Evidence | Lifetime Risk | Strength of Evidence | Lifetime Risk
Breast (female) | +++ | 55% to 65% | +++ | 45% to 47%
Ovary, fallopian tube, peritoneum | +++ | 39% | +++ | 11% to 17%
Breast (male) | + | 1% to 2% | +++ | 5% to 10%
Pancreas | ++ | Lower than BRCA2 | +++ | 3% to 5%
Prostate^a^ | + | Undefined | +++ | 27%

^a^For more information on the association between BRCA1/BRCA2 and prostate cancer, see the BRCA1 and BRCA2 section in Genetics of Prostate Cancer.

+++ Multiple studies demonstrated association and are relatively consistent.

++ Multiple studies and the predominance of the evidence are positive.

+ May be an association, predominantly single studies; smaller limited studies and/or inconsistent but weighted toward positive.

The risk to develop both breast and ovarian cancers is consistently higher in BRCA1 pathogenic variant carriers than in BRCA2 pathogenic variant carriers.[7,8] While the average penetrances of breast cancer and ovarian cancer in BRCA1/2 carriers may not be as high as initially estimated, they are substantial, both in relative and absolute terms, particularly in women born after 1940.[10-12]

Table 2. Estimated Cumulative Breast and Ovarian Cancer Risks in Carriers of BRCA1 and BRCA2 Pathogenic Variants

Study | Breast Cancer Risk (95% CI) | | Ovarian Cancer Risk (95% CI)
| BRCA1 | BRCA2 | BRCA1 | BRCA2
Antoniou et al. (2003) [7] | 65% (44–78)^a^ | 45% (31–56)^a^ | 39% (18–54)^a^ | 11% (2.4–19)^a^
Chen et al. (2007) [8] | 55% (50–59)^a^ | 47% (42–51)^a^ | 39% (34–45)^a^ | 17% (13–21)^a^
Kuchenbaecker et al. (2017) [13] | 72% (65–79)^b^ | 69% (61–77)^b^ | 44% (36–53)^b^ | 17% (11–25)^b^

CI = confidence interval.

^a^Risk estimate calculated up to age 70 years.

^b^Risk estimate calculated up to age 80 years.

### Female Breast Cancer Risks

#### First primary breast cancer risks

The estimated cumulative risks of breast cancer by age 70 years in two meta-analyses were 55% to 65% for carriers of BRCA1 pathogenic variants and 45% to 47% for carriers of BRCA2 pathogenic variants.[7,8] One of these studies provided prospective 10-year risks of developing cancer among asymptomatic carriers at various ages.[8] For more information, see Table 2.

#### Contralateral breast cancer (CBC) risk

Most studies that assess second primary breast cancer risk use CBCs, since it can be challenging to determine if ipsilateral breast cancers are recurrences or second primary breast cancers.

As early as 1995, the Breast Cancer Linkage Consortium estimated the risk of CBC in BRCA1 carriers to be as high as 60% by age 60 years.[14] More recent studies have confirmed an increased risk of CBC among both BRCA1 and BRCA2 carriers. Due to variability in study designs and populations studied, risk estimates vary considerably. The estimated cumulative 10-year risk for CBC ranges from 18.5% to 34.2% in BRCA1 carriers and from 10.8% to 29.9% in BRCA2 carriers.[15] Most studies report CBC rates exceeding 50% in BRCA1/BRCA2 carriers after 20 years of follow-up, which translates to a relatively constant incidence rate of 2% to 3% per year (which persists for at least 20 years).[16,17] The largest CBC study to date, the CARRIERS study, included 15,104 women. Results showed that after a median follow-up period of 11 years, BRCA1 carriers had a 2.7-fold increased rate of CBC when compared with noncarriers, and BRCA2 carriers had a 3.0-fold increased rate of CBC when compared with noncarriers.[18] The CBC risk was similar in women with estrogen receptor (ER)–positive and ER-negative cancers.

Several factors can increase CBC risk. These factors may help explain the variability of CBC rates observed in BRCA1/BRCA2 carriers:

- Age: Women whose first breast cancer was diagnosed at or before age 40 years have a significantly higher risk of developing a second breast cancer than women whose first breast cancer was diagnosed at a later age.[19]
- Family history: A family history of breast cancer, particularly in first- and/or second-degree relatives, is also associated with a significantly increased risk of CBC.
- Other genetics factors: The association between CBC risk and family history may be partially explained by other genetic factors. Data from the Consortium of Investigators of Modifiers of BRCA1/2 (CIMBA) have identified an association between CBC and polygenic risk scores (PRS) (which were based on 313 single nucleotide polymorphisms [SNPs] in this study).[15] Although the relative risks (RRs) for CBC were modest, they could have a strong influence on absolute risk, particularly in young women in whom the risks for CBC were the highest.

The following treatment options may have an impact on CBC risk in BRCA1/BRCA2 carriers:

- Chemotherapy: Research on homologous recombination pathway impairment in BRCA-related breast cancers suggests that chemotherapy regimens that cause double-stranded DNA breaks may reduce CBC risk by eliminating precancerous lesions in the contralateral breast. A large, Dutch cohort study found that BRCA1 carriers who were treated with chemotherapy had greater than a 50% reduction in CBCs when compared with those who did not receive chemotherapy.[20] A similar trend was seen in BRCA2 carriers, in which CBC risk reduction was greatest for women who received anthracycline- and taxane-based chemotherapies.
- Endocrine therapy: Retrospective data suggests that endocrine therapy has a protective effect when it is taken for primary breast cancer in BRCA1/BRCA2 carriers. However, these individuals still have a high absolute risk for CBC.[21]
- Radiation therapy: The Women’s Environmental Cancer and Radiation Epidemiology (WECARE) study did not find an elevated CBC risk among BRCA1/BRCA2 carriers treated with radiation therapy.[22]

Women who are planning their initial surgery for breast cancer treatment weigh the risks and benefits of risk-reducing bilateral mastectomy. During this process, factors that contribute to CBC risk may help optimize decision making when they are combined in a multifactorial risk model.

#### Breast cancer risks after ovarian cancer diagnosis

Key points:
- Treatment for ovarian cancer, namely oophorectomy and platinum-based chemotherapy, may confer protection against subsequent breast cancers.

Studies have explored the risk of primary breast cancer after BRCA-related ovarian cancer. In one study, 164 BRCA1/BRCA2 carriers with primary epithelial ovarian, fallopian tube, or primary peritoneal cancers were followed for subsequent events.[23] The risk of metachronous breast cancer at 5 years after a diagnosis of ovarian cancer was lower than previously reported for unaffected BRCA1/BRCA2 carriers. In this series, overall survival was dominated by ovarian cancer-related deaths. A similar study compared the risk of primary breast cancer in BRCA-related ovarian cancer patients and unaffected carriers.[24] The 2-year, 5-year, and 10-year risks of primary breast cancer were all statistically significantly lower in patients with ovarian cancer. The risk of CBC among women with a unilateral breast cancer before their ovarian cancer diagnosis was also lower than in women without ovarian cancer, although the difference did not reach statistical significance. These studies suggest that treatment for ovarian cancer, namely oophorectomy and platinum-based chemotherapy, may confer protection against subsequent breast cancers. In a single-institution cohort study of 364 patients with epithelial ovarian cancer who underwent BRCA pathogenic variant testing, 135 (37.1%) were found to carry a germline BRCA1 or BRCA2 pathogenic variant. Of the 135 BRCA1/BRCA2 carriers, 12 (8.9%) developed breast cancers. All breast cancers were stage 0 to stage II and diagnosed as follows: mammogram (7), palpable mass (3), and incidental finding during risk-reducing mastectomy (2). After a median follow-up period of 6.3 years, of the 12 patients with breast cancer after ovarian cancer, three died of recurrent ovarian cancer and one died of metastatic breast cancer.[25] Most of these cancers were detected with mammogram or clinical breast exam, suggesting that additional breast surveillance with other modalities or risk-reducing surgery may be of questionable value.

#### BRCA1/2-associated breast cancer pathology

Key point:
- Ductal carcinoma in situ (DCIS) is part of the spectrum of BRCA1/BRCA2-associated breast cancers, particularly in BRCA2 carriers.

Overall evidence suggests DCIS is part of the BRCA1/BRCA2 cancer spectrum, particularly in BRCA2 carriers. However, the prevalence of BRCA1/2 pathogenic variants in DCIS patients, unselected for family history, is less than 5%.[26,27]

There is growing evidence that preinvasive lesions are a component of the BRCA phenotype. The Breast Cancer Linkage Consortium initially reported a relative lack of an in situ component in BRCA1-associated breast cancers.[28] This has also been seen in two subsequent studies of BRCA1/BRCA2 carriers.[29,30] However, in a study of 369 DCIS cases, BRCA1 and BRCA2 pathogenic variants were detected in 0.8% and 2.4%, respectively, which is only slightly lower than previously reported prevalence in studies of invasive breast cancer patients.[26] A retrospective study of breast cancer cases in a high-risk clinic found similar rates of preinvasive lesions, particularly DCIS, among 73 BRCA-associated breast cancers and 146 pathogenic variant–negative cases.[31,32] A study of Ashkenazi Jewish (AJ) women, stratified by whether they were referred to a high-risk clinic or were unselected, showed similar prevalence of DCIS and invasive breast cancers in referred patients compared with one-third lower DCIS cases among unselected subjects.[27] Similarly, data about the prevalence of hyperplastic lesions have been inconsistent, with reports of increased [33,34] and decreased prevalence.[30] Similar to invasive breast cancer, DCIS diagnosed at an early age and/or with a family history of breast and/or ovarian cancer is more likely to be associated with a BRCA1/BRCA2 pathogenic variant.[35]

##### BRCA1-associated breast cancer pathology

Key point:
- Most BRCA1-associated breast cancers have triple negative and/or basal subtypes.

Several studies evaluating pathological patterns seen in BRCA1-associated breast cancers have suggested an association with adverse pathological and biological features. These findings include higher than expected frequencies of medullary histology, high histological grades, areas of necrosis, trabecular growth patterns, aneuploidy, high S-phase fractions, high mitotic indexes, and frequent TP53 variants.[28,36-42] In a large international series of 3,797 carriers of BRCA1 pathogenic variants, the median age at breast cancer diagnosis was 40 years.[42] Of breast tumors arising in BRCA1 carriers, 78% were ER-negative, 79% were progesterone receptor (PR)–negative, 90% were human epidermal growth factor two (HER2)–negative, and 69% were triple-negative. These findings were consistent with multiple smaller series.[38,43-46] In addition, the proportion of ER-negative tumors significantly decreased as the age at breast cancer diagnosis increased.[42]

There is considerable, but not complete, overlap between the triple-negative and basal-like subtype cancers, both of which are common in BRCA1-associated breast cancers,[47 ,48] particularly in women diagnosed before age 50 years.[45,49,50] A small proportion of BRCA1-related breast cancers are ER-positive, which are associated with later ages of onset.[51,52] These ER-positive cancers have clinical behavioral features that are intermediate between ER-negative BRCA1 cancers and ER-positive sporadic breast cancers, raising the possibility that there may be a unique mechanism by which they develop.

The prevalence of germline BRCA1 pathogenic variants in women with triple-negative breast cancer (TNBC) is significant, both in women undergoing clinical genetic testing (and thus, selected in large part for family history) and in unselected triple-negative patients, with pathogenic variants reported in 9% to 35%.[43,50,53-57] Notably, studies have demonstrated a high rate of BRCA1 pathogenic variants in unselected women with TNBC, particularly in those diagnosed before age 50 years. A large report of 1,824 patients with TNBC unselected for family history, recruited through 12 studies, identified 14.6% with a pathogenic variant in an inherited cancer susceptibility gene.[57] BRCA1 pathogenic variants accounted for the largest proportion (8.5%), followed by BRCA2 (2.7%); PALB2 (1.2%); and BARD1, RAD51D, RAD51C and BRIP1 (0.3%–0.5% for each gene). In this study, those with pathogenic variants in BRCA1/BRCA2 or other inherited cancer genes were diagnosed at an earlier age and had higher grade tumors than those without pathogenic variants. Specifically, among carriers of BRCA1 pathogenic variants, the average age at diagnosis was 44 years, and 94% had high-grade tumors. One study examined 308 individuals with TNBC. BRCA1 pathogenic variants were present in 45 of these individuals. Pathogenic variants were seen both in women unselected for family histories of breast cancer (11 of 58; 19%) and in those with family histories of breast cancer (26 of 111; 23%).[58] A meta-analysis based on 2,533 patients from 12 studies was conducted to assess the risk of a BRCA1 pathogenic variant in high-risk women with TNBC.[59] Results indicated that the RR of a BRCA1 pathogenic variant among women with versus without TNBC is 5.65 (95% CI, 4.15–7.69), and approximately two in nine women with triple-negative disease harbor a BRCA1 pathogenic variant. Interestingly, a study of 77 unselected patients with TNBC in which 15 (19.5%) had a germline pathogenic variant or somatic BRCA1/BRCA2 mutation demonstrated a lower risk of relapse in those with BRCA1 pathogenic variant–associated TNBC than in those with non-BRCA1-associated TNBC; this study was limited by its size.[54] A second study on BRCA1-associated versus non-BRCA1–associated TNBCs showed no differences in clinical outcomes between these groups. However, there was a trend toward more brain metastases in those with BRCA1-associated breast cancers. In both of these studies, all but one carrier of BRCA1 pathogenic variants received chemotherapy.[60] In contrast, HER2 positivity and young age at breast cancer diagnosis alone in the absence of family history or a second primary cancer does not increase the likelihood of a pathogenic variant in BRCA1, BRCA2, or TP53.[61]

It has been hypothesized that many BRCA1 tumors are derived from the basal epithelial layer of cells of the normal mammary gland, which account for 3% to 15% of unselected invasive ductal cancers. If the basal epithelial cells of the breast represent the breast stem cells, the regulatory role suggested for wild-type BRCA1 may partly explain the aggressive phenotype of BRCA1-associated breast cancer when BRCA1 function is damaged.[62] Further studies are needed to fully appreciate the significance of this subtype of breast cancer within the hereditary syndromes.

The most accurate method for identifying basal-like breast cancers is through gene expression studies, which have been used to classify breast cancers into biologically and clinically meaningful groups.[44,63,64] This technology has also been shown to correctly differentiate BRCA1- and BRCA2-associated tumors from sporadic tumors in a high proportion of cases.[65-67] Notably, among a set of breast tumors studied by gene expression array to determine molecular phenotype, all tumors with BRCA1 alterations fell within the basal tumor subtype;[44] however, this technology is not in routine use due to its high cost. Instead, immunohistochemical markers of basal epithelium have been proposed to identify basal-like breast cancers, which are typically negative for ER, PR, and HER2, and stain positive for cytokeratin 5/6, or epidermal growth factor receptor.[68-71] Based on these methods to measure protein expression, a number of studies have shown that most BRCA1-associated breast cancers are positive for basal epithelial markers.[38,45,70]

##### BRCA2-associated breast cancer pathology

Key point:
- Most BRCA2-associated breast cancers are hormone receptor (HR)–positive, although TNBCs are also overrepresented in BRCA2 carriers.

The phenotype for BRCA2-related tumors appears to be more heterogeneous and is less well-characterized than that of BRCA1, although they are generally ER- and PR-positive.[28,72,73] A large international series of 2,392 carriers of BRCA2 pathogenic variants found that only 23% of tumors arising in carriers of BRCA2 pathogenic variants were ER-negative; 36% were PR-negative; 87% were HER2-negative; and 16% were triple-negative.[42] A large report of 1,824 patients with TNBC unselected for family history, recruited through 12 studies, identified 2.7% with a BRCA2 pathogenic variant.[57] (Refer to the BRCA1-associated breast cancer pathology section of this summary for more information about this study.) A report from Iceland found less tubule formation, more nuclear pleomorphism, and higher mitotic rates in BRCA2-related tumors than in sporadic controls; however, a single BRCA2 founder pathogenic variant (999del5) accounts for nearly all hereditary breast cancer in this population, thus limiting the generalizability of this observation.[74] A large case series from North America and Europe described a greater proportion of BRCA2-associated tumors with continuous pushing margins (a histopathological description of a pattern of invasion), fewer tubules, and lower mitotic counts.[75] Other reports suggest that BRCA2-related tumors include an excess of lobular and tubulolobular histologies.[37,72] In summary, histological characteristics associated with BRCA2 pathogenic variants have been inconsistent.

### Ovarian, Fallopian Tube, and Primary Peritoneal Cancer Risks

Key points:
- Cumulative ovarian cancer risk is 39% in BRCA1 carriers and ranges from 11% to 17% in BRCA2 carriers.
- Having a BRCA1/BRCA2 pathogenic variant elevates risks for fallopian tube and primary peritoneal cancers. However, specific risks for these cancers are not yet known.

The estimated cumulative risks of ovarian cancer by age 70 years in two meta-analyses were 39% for carriers of BRCA1 pathogenic variants and 11% to 17% for carriers of BRCA2 pathogenic variants.[7,8] One of these studies provided prospective 10-year risks of developing cancer among asymptomatic carriers at various ages.[8]

BRCA pathogenic variants also confer an increased risk of fallopian tube and primary peritoneal carcinomas. One large study from a familial registry of carriers of BRCA1 pathogenic variants has found a 120-fold RR of fallopian tube cancer among carriers of BRCA1 pathogenic variants compared with the general population.[2] The risk of primary peritoneal cancer among carriers of BRCA pathogenic variants with intact ovaries is increased but remains poorly quantified, despite a residual risk of 3% to 4% 20 years after risk-reducing salpingo-oophorectomy.[76,77] A study of 108 women with fallopian tube cancer identified pathogenic variants in 55.6% of the Jewish women and 26.4% of non-Jewish women (30.6% overall).[78] Estimates of the frequency of fallopian tube cancer in carriers of BRCA pathogenic variants are limited by the lack of precision in the assignment of site of origin for high-grade, metastatic, serous carcinomas at initial presentation.[2,78-80]

#### Pathologies of BRCA1/2-associated ovarian, fallopian tube, and primary peritoneal cancers

Key points:
- BRCA1/2-associated ovarian cancers are more likely to have high-grade serous adenocarcinoma histologies.
- Occult lesions found in the fallopian tubes of BRCA carriers suggest that many BRCA-associated ovarian cancers may originate in the fallopian tubes.

Ovarian cancers in women with BRCA1 and BRCA2 pathogenic variants are more likely to be high-grade serous adenocarcinomas and are less likely to be mucinous or borderline tumors.[81-85] Fallopian tube cancers and peritoneal carcinomas are also part of the BRCA-associated disease spectrum.[79,86]

Histopathological examinations of fallopian tubes removed from women with a hereditary predisposition to ovarian cancer show dysplastic and hyperplastic lesions that are suggestive of a premalignant phenotype.[87,88] Occult carcinomas have been reported in 2% to 11% of adnexa removed from carriers of BRCA pathogenic variants at the time of risk-reducing surgery.[89-91] Most of these occult lesions are seen in the fallopian tubes, which has led to the hypothesis that many BRCA-associated ovarian cancers may actually have originated in the fallopian tubes. Specifically, the distal segment of the fallopian tubes (containing the fimbriae) has been implicated as a common origin of the high-grade serous cancers seen in BRCA pathogenic variant carriers, based on the close proximity of the fimbriae to the ovarian surface, exposure of the fimbriae to the peritoneal cavity, and the broad surface area in the fimbriae.[92] Because of the multicentric origin of high-grade serous carcinomas from Müllerian-derived tissue, staging of ovarian, tubal, and peritoneal carcinomas is now considered collectively by the International Federation of Gynecology and Obstetrics. The term high-grade serous ovarian carcinoma may be used to represent high-grade pelvic serous carcinoma for consistency in language.[93]

High-grade serous ovarian carcinomas have a higher incidence of somatic TP53 variants.[81,94] DNA microarray technology suggests distinct molecular pathways of carcinogenesis between BRCA1, BRCA2, and sporadic ovarian cancers.[95] Furthermore, data suggest that BRCA-related ovarian cancers metastasize more frequently to the viscera, while sporadic ovarian cancers remain confined to the peritoneum.[96]

Unlike high-grade serous carcinomas, low-grade serous ovarian cancers are less likely to be part of the BRCA1/BRCA2 spectrum.[97,98]

### Uterine Cancer Risk

Key point:
- Serous uterine cancer risk may be elevated in BRCA1 carriers who used tamoxifen. However, there is mixed evidence on this topic.

Some reports have suggested an increased incidence of uterine carcinoma in BRCA1/2 pathogenic variant carriers,[99] whereas others have not confirmed an elevated risk of serous uterine cancer.[100] A prospective study of 857 women suggested that any increased incidence of uterine cancer appeared to be among carriers of BRCA1 pathogenic variants who used tamoxifen;[101] this was confirmed by the same group in a later study of 4,456 carriers of BRCA1/BRCA2 pathogenic variants.[102] Even with tamoxifen use, the excess risk of endometrial cancer was small, with a 10-year cumulative risk of 2%.[102] In addition, the use of tamoxifen can now be minimized, given the options of raloxifene (which does not increase the risk of uterine cancer) and aromatase inhibitors for breast cancer prevention in postmenopausal women.

### Male Breast Cancer Risk

Men with BRCA2 pathogenic variants, and to a lesser extent BRCA1 pathogenic variants, have an increased risk to develop breast cancer, with lifetime risks ranging from 5% to 10% and 1% to 2%, respectively.[2,3,9,103,104]

### Prostate Cancer Risk

Key points:
- BRCA2 carriers have up to a sevenfold increased risk of developing prostate cancer when compared with individuals in the general population.
- BRCA2-associated prostate cancers are more likely to be aggressive than sporadic prostate cancers.

Men carrying BRCA2 pathogenic variants, and to a lesser extent BRCA1 pathogenic variants, have an approximately threefold to sevenfold increased risk of developing prostate cancer.[1,3,5,6,9,105-108] BRCA2-associated prostate cancers also appear to be more aggressive than sporadic prostate cancers.[109-114] For more information, see the BRCA1 and BRCA2 section in Genetics of Prostate Cancer.

### Pancreatic Cancer Risk

Key point:
- The lifetime risk of pancreatic cancer in BRCA2 carriers is estimated to be 3% to 5%, with lower risks in BRCA1 carriers.

Studies of familial pancreatic cancer (FPC) [115-119] and unselected series of pancreatic cancer [120-122] have also supported an association with BRCA2, and to a lesser extent, BRCA1.[5] Overall, it appears that between 3% to 15% of families with FPC may have germline BRCA2 pathogenic variants, with pancreatic cancer risk increasing as individuals have a greater number of affected relatives.[115-117] Similarly, studies of unselected pancreatic cancers have reported BRCA2 pathogenic variant frequencies between 3% to 7%, with these numbers approaching 10% in individuals of AJ descent.[120,121,123] The lifetime risk of pancreatic cancer in BRCA2 carriers is estimated to be 3% to 5%,[1,3,9] compared with an estimated lifetime risk of 0.5% by age 70 years in the general population.[124] A large, single-institution study of more than 1,000 carriers of pathogenic variants found a 21-fold increased risk of pancreatic cancer among BRCA2 carriers and a 4.7-fold increased risk among carriers of BRCA1 pathogenic variants, compared with incidence in the general population.[108]

### Melanoma Risk

Melanoma is another cancer that is associated with BRCA2 pathogenic variants in some, but not all, studies.[1] It is unclear if BRCA1 and BRCA2 pathogenic variants increase melanoma risk based on the current evidence.[125,126] For more information, see the BRCA1 and BRCA2 section in Genetics of Skin Cancer.

### Other Cancer Risks

Taken together, there are insufficient data to support an increased risk of colorectal cancer (CRC) in BRCA1 and BRCA2 carriers. Therefore, at this time, carriers of BRCA1 pathogenic variants should adhere to population-screening recommendations for CRC.[2-5,105,127-134]

There is mounting evidence supporting an association between BRCA1/BRCA2 pathogenic variants and increased gastric cancer risk. Multigene panel testing of over 80 genes (hereditary cancer syndrome genes, including hereditary gastric cancer) in 34 patients with gastric cancer demonstrated that six patients had a pathogenic variant (17.6%), half of which were pathogenic variants in BRCA1/BRCA2.[135] In a similar study, 515 patients with esophagogastric cancers participated in genetic testing that searched for pathogenic variants in up to 88 hereditary cancer syndrome genes. Results indicated that 48 of 243 patients with gastric cancer (19.8%) had a pathogenic variant in one of these genes.[136] Twelve patients with either a gastric cancer or a gastroesophageal junction cancer had a BRCA1/BRCA2 pathogenic variant. Incidences of 26 cancers in a group of 3,184 BRCA1 and 2,157 BRCA2 families were compared with the incidences of these cancers in the general population and were matched by age, country, birth cohort, and RRs (which were equivalent to standardized incidence ratios).[9] The RRs of developing gastric cancer were 2.17 and 3.69 in BRCA1 and BRCA2 carriers, respectively. Furthermore, female BRCA2 carriers had a RR of 6.89 for developing gastric cancer, while male BRCA2 carriers had a RR of 2.76 for developing gastric cancer. Studies have demonstrated that gastric cancers in patients with BRCA1/BRCA2 pathogenic variants have mutational signatures consistent with defects in DNA double-stranded break repair (via homologous recombination). This provides biological plausibility for the link between gastric cancer and BRCA1/BRCA2 pathogenic variants.[137,138] On the contrary, a meta-analysis of five studies did not find an association between BRCA1 pathogenic variants and increased gastric cancer risk (RR, 1.70; 95% CI, 0.93–3.09). However, this meta-analysis did find an association between BRCA2 pathogenic variants and increased gastric cancer risk over six studies (RR, 2.15; 95% CI, 1.98–2.33).[139] Taken together, these data suggest that there is an association between BRCA2 pathogenic variants and gastric cancer risk and a possible association between BRCA1 pathogenic variants and gastric cancer risk. Currently, gastric cancer screening is not indicated for BRCA1/BRCA2 carriers.

### Risk Modifiers

The observed variation in penetrance has led to the hypothesis that other genetic and/or environmental factors modify cancer risk in carriers of BRCA1/2 pathogenic variants. There is a growing body of literature identifying genetic and nongenetic factors that contribute to the observed variation in cancer rates seen in families with BRCA1/BRCA2 pathogenic variants.

#### Genetic modifiers

The largest studies investigating genetic modifiers of breast and ovarian cancer risk to date have come from the CIMBA, a large international effort with genotypic and phenotypic data on more than 15,000 BRCA1 and 10,000 BRCA2 carriers.[140] Using candidate gene analysis and genome-wide association studies, CIMBA has identified several loci associated both with increased and decreased risks of breast cancer and ovarian cancer. Some of the single nucleotide variants (SNVs) are related to subtypes of breast cancer, such as HR and HER2/neu statuses. The risks conferred are all modest but if operating in a multiplicative fashion could significantly impact risk of cancer in carriers of BRCA1/BRCA2 pathogenic variants. Currently, clinicians do not test for SNVs, and they are not currently being used in clinical decision making.

#### Lifestyle factors, reproductive factors, and other modifiers of cancer risks

For more information about risk factors that may increase cancer risks in BRCA1/2 carriers, see the following sections in the Genetics of Breast and Gynecologic Cancers summary:

- Risk Factors for Breast Cancer
- Risk Factors for Ovarian Cancer

### Genotype-Phenotype Correlations

Some genotype-phenotype correlations have been identified in both BRCA1 and BRCA2 pathogenic variant families. None of the studies have had sufficient numbers of pathogenic variant–positive individuals to make definitive conclusions, and the findings are probably not sufficiently established to use in individual risk assessment and management. Studies have identified ovarian cancer cluster regions and breast cancer cluster regions in BRCA1 and BRCA2.[141- 144 ,7,145- 148] Data from CIMBA also found breast cancer cluster regions and ovarian cancer cluster regions in both genes. The data, which consisted of 19,581 BRCA1 pathogenic variant carriers and 11,900 BRCA2 pathogenic variant carriers, were analyzed to estimate hazard ratios (HRs) for breast cancer and ovarian cancer by pathogenic variant type, function, and nucleotide position.[149] Incidence of breast cancer, incidence of ovarian cancer, and age at diagnosis differed by variant class. Further evaluation of these findings is needed before they can be translated into clinical practice.

In an Australian study of 122 families with a pathogenic variant in BRCA1, large genomic rearrangement variants were associated with higher-risk features in breast and ovarian cancers, including younger age at breast cancer diagnosis and higher incidence of bilateral breast cancers.[150]

Studies of penetrance for carriers of specific individual variants are not usually large enough to provide stable estimates, but numerous studies of the AJ founder pathogenic variants have been conducted. One group of researchers analyzed the subset of families with one of the AJ founder pathogenic variants from its larger meta-analyses and found that the estimated penetrance for the individual pathogenic variants was very similar to the corresponding estimates among all carriers.[151] A later study of 4,649 women with BRCA pathogenic variants reported significantly lower RRs for breast cancer in those with the BRCA2 6174delT variant than in those with other BRCA2 variants (HR, 0.35; 95% confidence interval [CI], 0.18–0.69).[152]

Another study from the CIMBA group looked at the phenotype of women with breast cancer who had inherited pathogenic variants in both BRCA1 and BRCA2.[153] The majority of women in this study carried common AJ pathogenic variants. Compared with women who were heterozygous for the same pathogenic variant (heterozygote controls), women who were heterozygous for both BRCA1 and BRCA2 were more likely to be diagnosed with breast cancer than women who were heterozygote controls, and more likely to be diagnosed with ovarian cancer than women who were heterozygote controls with BRCA2, but not those with BRCA1 pathogenic variants. Similarly, age at breast cancer onset was younger in carriers of both variants compared with women who were heterozygote controls with BRCA2, but not compared with those with BRCA1 pathogenic variants. The percentage of women with both variants and ER-positive and PR-positive breast cancers was intermediate between the heterozygote controls with BRCA1 pathogenic variants and those with BRCA2 pathogenic variants. The authors concluded that women who inherit pathogenic variants in both BRCA1 and BRCA2 may be managed similarly to carriers of only a BRCA1 variant.

### References

Cancer risks in BRCA2 mutation carriers. The Breast Cancer Linkage Consortium. J Natl Cancer Inst 91 (15): 1310-6, 1999.10433620 99362511
Brose MS, Rebbeck TR, Calzone KA, et al.: Cancer risk estimates for BRCA1 mutation carriers identified in a risk evaluation program. J Natl Cancer Inst 94 (18): 1365-72, 2002.12237282 22222646
Risch HA, McLaughlin JR, Cole DE, et al.: Population BRCA1 and BRCA2 mutation frequencies and cancer penetrances: a kin-cohort study in Ontario, Canada. J Natl Cancer Inst 98 (23): 1694-706, 2006.17148771
Struewing JP, Hartge P, Wacholder S, et al.: The risk of cancer associated with specific mutations of BRCA1 and BRCA2 among Ashkenazi Jews. N Engl J Med 336 (20): 1401-8, 1997.9145676 97274028
Thompson D, Easton DF; Breast Cancer Linkage Consortium: Cancer Incidence in BRCA1 mutation carriers. J Natl Cancer Inst 94 (18): 1358-65, 2002.12237281 22222645
van Asperen CJ, Brohet RM, Meijers-Heijboer EJ, et al.: Cancer risks in BRCA2 families: estimates for sites other than breast and ovary. J Med Genet 42 (9): 711-9, 2005.16141007
Antoniou A, Pharoah PD, Narod S, et al.: Average risks of breast and ovarian cancer associated with BRCA1 or BRCA2 mutations detected in case Series unselected for family history: a combined analysis of 22 studies. Am J Hum Genet 72 (5): 1117-30, 2003.12677558 22589965
Chen S, Parmigiani G: Meta-analysis of BRCA1 and BRCA2 penetrance. J Clin Oncol 25 (11): 1329-33, 2007.17416853
Li S, Silvestri V, Leslie G, et al.: Cancer Risks Associated With BRCA1 and BRCA2 Pathogenic Variants. J Clin Oncol 40 (14): 1529-1541, 2022.35077220
King MC, Marks JH, Mandell JB, et al.: Breast and ovarian cancer risks due to inherited mutations in BRCA1 and BRCA2. Science 302 (5645): 643-6, 2003.14576434 22938359
Litton JK, Ready K, Chen H, et al.: Earlier age of onset of BRCA mutation-related cancers in subsequent generations. Cancer 118 (2): 321-5, 2012.21913181
Gabai-Kapara E, Lahad A, Kaufman B, et al.: Population-based screening for breast and ovarian cancer risk due to BRCA1 and BRCA2. Proc Natl Acad Sci U S A 111 (39): 14205-10, 2014.25192939
Kuchenbaecker KB, Hopper JL, Barnes DR, et al.: Risks of Breast, Ovarian, and Contralateral Breast Cancer for BRCA1 and BRCA2 Mutation Carriers. JAMA 317 (23): 2402-2416, 2017.28632866
Easton DF, Ford D, Bishop DT: Breast and ovarian cancer incidence in BRCA1-mutation carriers. Breast Cancer Linkage Consortium. Am J Hum Genet 56 (1): 265-71, 1995.7825587 95126121
Lakeman IMM, van den Broek AJ, Vos JAM, et al.: The predictive ability of the 313 variant-based polygenic risk score for contralateral breast cancer risk prediction in women of European ancestry with a heterozygous BRCA1 or BRCA2 pathogenic variant. Genet Med 23 (9): 1726-1737, 2021.34113011
Pierce LJ, Phillips KA, Griffith KA, et al.: Local therapy in BRCA1 and BRCA2 mutation carriers with operable breast cancer: comparison of breast conservation and mastectomy. Breast Cancer Res Treat 121 (2): 389-98, 2010.20411323
Basu NN, Ingham S, Hodson J, et al.: Risk of contralateral breast cancer in BRCA1 and BRCA2 mutation carriers: a 30-year semi-prospective analysis. Fam Cancer 14 (4): 531-8, 2015.26239694
Yadav S, Boddicker NJ, Na J, et al.: Contralateral Breast Cancer Risk Among Carriers of Germline Pathogenic Variants in ATM, BRCA1, BRCA2, CHEK2, and PALB2. J Clin Oncol 41 (9): 1703-1713, 2023.36623243
Su L, Xu Y, Ouyang T, et al.: Contralateral breast cancer risk in BRCA1 and BRCA2 mutation carriers in a large cohort of unselected Chinese breast cancer patients. Int J Cancer 146 (12): 3335-3342, 2020.32037537
Akdeniz D, van Barele M, Heemskerk-Gerritsen BAM, et al.: Effects of chemotherapy on contralateral breast cancer risk in BRCA1 and BRCA2 mutation carriers: A nationwide cohort study. Breast 61: 98-107, 2022.34929424
Evron E, Ben-David MA, Kaidar-Person O, et al.: Nonsurgical Options for Risk Reduction of Contralateral Breast Cancer in BRCA Mutation Carriers With Early-Stage Breast Cancer. J Clin Oncol 41 (5): 964-969, 2023.36306484
Reiner AS, Robson ME, Mellemkjær L, et al.: Radiation Treatment, ATM, BRCA1/2, and CHEK2*1100delC Pathogenic Variants and Risk of Contralateral Breast Cancer. J Natl Cancer Inst 112 (12): 1275-1279, 2020.32119081
Domchek SM, Jhaveri K, Patil S, et al.: Risk of metachronous breast cancer after BRCA mutation-associated ovarian cancer. Cancer 119 (7): 1344-8, 2013.23165893
Vencken PM, Kriege M, Hooning M, et al.: The risk of primary and contralateral breast cancer after ovarian cancer in BRCA1/BRCA2 mutation carriers: Implications for counseling. Cancer 119 (5): 955-62, 2013.23165859
Gangi A, Cass I, Paik D, et al.: Breast cancer following ovarian cancer in BRCA mutation carriers. JAMA Surg 149 (12): 1306-13, 2014.25372568
Claus EB, Petruzella S, Matloff E, et al.: Prevalence of BRCA1 and BRCA2 mutations in women diagnosed with ductal carcinoma in situ. JAMA 293 (8): 964-9, 2005.15728167
Smith KL, Adank M, Kauff N, et al.: BRCA mutations in women with ductal carcinoma in situ. Clin Cancer Res 13 (14): 4306-10, 2007.17634561
Pathology of familial breast cancer: differences between breast cancers in carriers of BRCA1 or BRCA2 mutations and sporadic cases. Breast Cancer Linkage Consortium. Lancet 349 (9064): 1505-10, 1997.9167459 97310292
Hwang ES, McLennan JL, Moore DH, et al.: Ductal carcinoma in situ in BRCA mutation carriers. J Clin Oncol 25 (6): 642-7, 2007.17210933
Adem C, Reynolds C, Soderberg CL, et al.: Pathologic characteristics of breast parenchyma in patients with hereditary breast carcinoma, including BRCA1 and BRCA2 mutation carriers. Cancer 97 (1): 1-11, 2003.12491499
Arun B, Vogel KJ, Lopez A, et al.: High prevalence of preinvasive lesions adjacent to BRCA1/2-associated breast cancers. Cancer Prev Res (Phila Pa) 2 (2): 122-7, 2009.19174581
Garber JE: BRCA1/2-associated and sporadic breast cancers: fellow travelers or not? Cancer Prev Res (Phila Pa) 2 (2): 100-3, 2009.19174575
Hoogerbrugge N, Bult P, Bonenkamp JJ, et al.: Numerous high-risk epithelial lesions in familial breast cancer. Eur J Cancer 42 (15): 2492-8, 2006.16908132
Kauff ND, Brogi E, Scheuer L, et al.: Epithelial lesions in prophylactic mastectomy specimens from women with BRCA mutations. Cancer 97 (7): 1601-8, 2003.12655515
Hall MJ, Reid JE, Wenstrup RJ: Prevalence of BRCA1 and BRCA2 mutations in women with breast carcinoma In Situ and referred for genetic testing. Cancer Prev Res (Phila) 3 (12): 1579-85, 2010.21149333
Eisinger F, Jacquemier J, Charpin C, et al.: Mutations at BRCA1: the medullary breast carcinoma revisited. Cancer Res 58 (8): 1588-92, 1998.9563465 98222929
Armes JE, Egan AJ, Southey MC, et al.: The histologic phenotypes of breast carcinoma occurring before age 40 years in women with and without BRCA1 or BRCA2 germline mutations: a population-based study. Cancer 83 (11): 2335-45, 1998.9840533 99054268
Foulkes WD, Stefansson IM, Chappuis PO, et al.: Germline BRCA1 mutations and a basal epithelial phenotype in breast cancer. J Natl Cancer Inst 95 (19): 1482-5, 2003.14519755
Verhoog LC, Brekelmans CT, Seynaeve C, et al.: Survival and tumour characteristics of breast-cancer patients with germline mutations of BRCA1. Lancet 351 (9099): 316-21, 1998.9652611 98314719
Manié E, Vincent-Salomon A, Lehmann-Che J, et al.: High frequency of TP53 mutation in BRCA1 and sporadic basal-like carcinomas but not in BRCA1 luminal breast tumors. Cancer Res 69 (2): 663-71, 2009.19147582
Southey MC, Ramus SJ, Dowty JG, et al.: Morphological predictors of BRCA1 germline mutations in young women with breast cancer. Br J Cancer 104 (6): 903-9, 2011.21343941
Mavaddat N, Barrowdale D, Andrulis IL, et al.: Pathology of breast and ovarian cancers among BRCA1 and BRCA2 mutation carriers: results from the Consortium of Investigators of Modifiers of BRCA1/2 (CIMBA). Cancer Epidemiol Biomarkers Prev 21 (1): 134-47, 2012.22144499
Lakhani SR, Van De Vijver MJ, Jacquemier J, et al.: The pathology of familial breast cancer: predictive value of immunohistochemical markers estrogen receptor, progesterone receptor, HER-2, and p53 in patients with mutations in BRCA1 and BRCA2. J Clin Oncol 20 (9): 2310-8, 2002.11981002 21977733
Sorlie T, Tibshirani R, Parker J, et al.: Repeated observation of breast tumor subtypes in independent gene expression data sets. Proc Natl Acad Sci U S A 100 (14): 8418-23, 2003.12829800
Lakhani SR, Reis-Filho JS, Fulford L, et al.: Prediction of BRCA1 status in patients with breast cancer using estrogen receptor and basal phenotype. Clin Cancer Res 11 (14): 5175-80, 2005.16033833
Lee E, McKean-Cowdin R, Ma H, et al.: Characteristics of triple-negative breast cancer in patients with a BRCA1 mutation: results from a population-based study of young women. J Clin Oncol 29 (33): 4373-80, 2011.22010008
Anders C, Carey LA: Understanding and treating triple-negative breast cancer. Oncology (Williston Park) 22 (11): 1233-9; discussion 1239-40, 1243, 2008.18980022
Atchley DP, Albarracin CT, Lopez A, et al.: Clinical and pathologic characteristics of patients with BRCA-positive and BRCA-negative breast cancer. J Clin Oncol 26 (26): 4282-8, 2008.18779615
Kwon JS, Gutierrez-Barrera AM, Young D, et al.: Expanding the criteria for BRCA mutation testing in breast cancer survivors. J Clin Oncol 28 (27): 4214-20, 2010.20733129
Young SR, Pilarski RT, Donenberg T, et al.: The prevalence of BRCA1 mutations among young women with triple-negative breast cancer. BMC Cancer 9: 86, 2009.19298662
Tung N, Wang Y, Collins LC, et al.: Estrogen receptor positive breast cancers in BRCA1 mutation carriers: clinical risk factors and pathologic features. Breast Cancer Res 12 (1): R12, 2010.20149218
Lakhani SR, Khanna KK, Chenevix-Trench G: Are estrogen receptor-positive breast cancers in BRCA1 mutation carriers sporadic? Breast Cancer Res 12 (2): 104, 2010.20346095
Foulkes WD, Metcalfe K, Sun P, et al.: Estrogen receptor status in BRCA1- and BRCA2-related breast cancer: the influence of age, grade, and histological type. Clin Cancer Res 10 (6): 2029-34, 2004.15041722
Gonzalez-Angulo AM, Timms KM, Liu S, et al.: Incidence and outcome of BRCA mutations in unselected patients with triple receptor-negative breast cancer. Clin Cancer Res 17 (5): 1082-9, 2011.21233401
Rummel S, Varner E, Shriver CD, et al.: Evaluation of BRCA1 mutations in an unselected patient population with triple-negative breast cancer. Breast Cancer Res Treat 137 (1): 119-25, 2013.23192404
Greenup R, Buchanan A, Lorizio W, et al.: Prevalence of BRCA mutations among women with triple-negative breast cancer (TNBC) in a genetic counseling cohort. Ann Surg Oncol 20 (10): 3254-8, 2013.23975317
Couch FJ, Hart SN, Sharma P, et al.: Inherited mutations in 17 breast cancer susceptibility genes among a large triple-negative breast cancer cohort unselected for family history of breast cancer. J Clin Oncol 33 (4): 304-11, 2015.25452441
Robertson L, Hanson H, Seal S, et al.: BRCA1 testing should be offered to individuals with triple-negative breast cancer diagnosed below 50 years. Br J Cancer 106 (6): 1234-8, 2012.22333603
Tun NM, Villani G, Ong K, et al.: Risk of having BRCA1 mutation in high-risk women with triple-negative breast cancer: a meta-analysis. Clin Genet 85 (1): 43-8, 2014.24000781
Lee LJ, Alexander B, Schnitt SJ, et al.: Clinical outcome of triple negative breast cancer in BRCA1 mutation carriers and noncarriers. Cancer 117 (14): 3093-100, 2011.21264845
Eccles DM, Li N, Handwerker R, et al.: Genetic testing in a cohort of young patients with HER2-amplified breast cancer. Ann Oncol 27 (3): 467-73, 2016.26681682
Foulkes WD: BRCA1 functions as a breast stem cell regulator. J Med Genet 41 (1): 1-5, 2004.14729816
Perou CM, Sørlie T, Eisen MB, et al.: Molecular portraits of human breast tumours. Nature 406 (6797): 747-52, 2000.10963602
Sørlie T, Perou CM, Tibshirani R, et al.: Gene expression patterns of breast carcinomas distinguish tumor subclasses with clinical implications. Proc Natl Acad Sci U S A 98 (19): 10869-74, 2001.11553815
Hedenfalk I, Duggan D, Chen Y, et al.: Gene-expression profiles in hereditary breast cancer. N Engl J Med 344 (8): 539-48, 2001.11207349
Wessels LF, van Welsem T, Hart AA, et al.: Molecular classification of breast carcinomas by comparative genomic hybridization: a specific somatic genetic profile for BRCA1 tumors. Cancer Res 62 (23): 7110-7, 2002.12460933
Palacios J, Honrado E, Osorio A, et al.: Immunohistochemical characteristics defined by tissue microarray of hereditary breast cancer not attributable to BRCA1 or BRCA2 mutations: differences from breast carcinomas arising in BRCA1 and BRCA2 mutation carriers. Clin Cancer Res 9 (10 Pt 1): 3606-14, 2003.14506147
Nielsen TO, Hsu FD, Jensen K, et al.: Immunohistochemical and clinical characterization of the basal-like subtype of invasive breast carcinoma. Clin Cancer Res 10 (16): 5367-74, 2004.15328174
Palacios J, Honrado E, Osorio A, et al.: Phenotypic characterization of BRCA1 and BRCA2 tumors based in a tissue microarray study with 37 immunohistochemical markers. Breast Cancer Res Treat 90 (1): 5-14, 2005.15770521
Laakso M, Loman N, Borg A, et al.: Cytokeratin 5/14-positive breast cancer: true basal phenotype confined to BRCA1 tumors. Mod Pathol 18 (10): 1321-8, 2005.15990899
Cheang MC, Voduc D, Bajdik C, et al.: Basal-like breast cancer defined by five biomarkers has superior prognostic value than triple-negative phenotype. Clin Cancer Res 14 (5): 1368-76, 2008.18316557
Marcus JN, Watson P, Page DL, et al.: Hereditary breast cancer: pathobiology, prognosis, and BRCA1 and BRCA2 gene linkage. Cancer 77 (4): 697-709, 1996.8616762 96186854
Marcus JN, Watson P, Page DL, et al.: BRCA2 hereditary breast cancer pathophenotype. Breast Cancer Res Treat 44 (3): 275-7, 1997.9266108
Agnarsson BA, Jonasson JG, Björnsdottir IB, et al.: Inherited BRCA2 mutation associated with high grade breast cancer. Breast Cancer Res Treat 47 (2): 121-7, 1998.9497100 98156832
Lakhani SR, Jacquemier J, Sloane JP, et al.: Multifactorial analysis of differences between sporadic breast cancers and cancers involving BRCA1 and BRCA2 mutations. J Natl Cancer Inst 90 (15): 1138-45, 1998.9701363
Casey MJ, Synder C, Bewtra C, et al.: Intra-abdominal carcinomatosis after prophylactic oophorectomy in women of hereditary breast ovarian cancer syndrome kindreds associated with BRCA1 and BRCA2 mutations. Gynecol Oncol 97 (2): 457-67, 2005.15863145
Finch A, Beiner M, Lubinski J, et al.: Salpingo-oophorectomy and the risk of ovarian, fallopian tube, and peritoneal cancers in women with a BRCA1 or BRCA2 Mutation. JAMA 296 (2): 185-92, 2006.16835424
Vicus D, Finch A, Cass I, et al.: Prevalence of BRCA1 and BRCA2 germ line mutations among women with carcinoma of the fallopian tube. Gynecol Oncol 118 (3): 299-302, 2010.20570322
Levine DA, Argenta PA, Yee CJ, et al.: Fallopian tube and primary peritoneal carcinomas associated with BRCA mutations. J Clin Oncol 21 (22): 4222-7, 2003.14615451
Aziz S, Kuperstein G, Rosen B, et al.: A genetic epidemiological study of carcinoma of the fallopian tube. Gynecol Oncol 80 (3): 341-5, 2001.11263928
Lakhani SR, Manek S, Penault-Llorca F, et al.: Pathology of ovarian cancers in BRCA1 and BRCA2 carriers. Clin Cancer Res 10 (7): 2473-81, 2004.15073127
Evans DG, Young K, Bulman M, et al.: Probability of BRCA1/2 mutation varies with ovarian histology: results from screening 442 ovarian cancer families. Clin Genet 73 (4): 338-45, 2008.18312450
Tonin PN, Maugard CM, Perret C, et al.: A review of histopathological subtypes of ovarian cancer in BRCA-related French Canadian cancer families. Fam Cancer 6 (4): 491-7, 2007.17636423
Bolton KL, Chenevix-Trench G, Goh C, et al.: Association between BRCA1 and BRCA2 mutations and survival in women with invasive epithelial ovarian cancer. JAMA 307 (4): 382-90, 2012.22274685
Liu J, Cristea MC, Frankel P, et al.: Clinical characteristics and outcomes of BRCA-associated ovarian cancer: genotype and survival. Cancer Genet 205 (1-2): 34-41, 2012 Jan-Feb.22429596
Crum CP, Drapkin R, Kindelberger D, et al.: Lessons from BRCA: the tubal fimbria emerges as an origin for pelvic serous cancer. Clin Med Res 5 (1): 35-44, 2007.17456833
Piek JM, van Diest PJ, Zweemer RP, et al.: Dysplastic changes in prophylactically removed Fallopian tubes of women predisposed to developing ovarian cancer. J Pathol 195 (4): 451-6, 2001.11745677
Carcangiu ML, Radice P, Manoukian S, et al.: Atypical epithelial proliferation in fallopian tubes in prophylactic salpingo-oophorectomy specimens from BRCA1 and BRCA2 germline mutation carriers. Int J Gynecol Pathol 23 (1): 35-40, 2004.14668548
Mehra K, Mehrad M, Ning G, et al.: STICS, SCOUTs and p53 signatures; a new language for pelvic serous carcinogenesis. Front Biosci (Elite Ed) 3: 625-34, 2011.21196340
Powell CB, Chen LM, McLennan J, et al.: Risk-reducing salpingo-oophorectomy (RRSO) in BRCA mutation carriers: experience with a consecutive series of 111 patients using a standardized surgical-pathological protocol. Int J Gynecol Cancer 21 (5): 846-51, 2011.21670699
Finch A, Shaw P, Rosen B, et al.: Clinical and pathologic findings of prophylactic salpingo-oophorectomies in 159 BRCA1 and BRCA2 carriers. Gynecol Oncol 100 (1): 58-64, 2006.16137750
Medeiros F, Muto MG, Lee Y, et al.: The tubal fimbria is a preferred site for early adenocarcinoma in women with familial ovarian cancer syndrome. Am J Surg Pathol 30 (2): 230-6, 2006.16434898
Prat J; FIGO Committee on Gynecologic Oncology: Staging classification for cancer of the ovary, fallopian tube, and peritoneum. Int J Gynaecol Obstet 124 (1): 1-5, 2014.24219974
Schorge JO, Muto MG, Lee SJ, et al.: BRCA1-related papillary serous carcinoma of the peritoneum has a unique molecular pathogenesis. Cancer Res 60 (5): 1361-4, 2000.10728699
Jazaeri AA, Yee CJ, Sotiriou C, et al.: Gene expression profiles of BRCA1-linked, BRCA2-linked, and sporadic ovarian cancers. J Natl Cancer Inst 94 (13): 990-1000, 2002.12096084
Gourley C, Michie CO, Roxburgh P, et al.: Increased incidence of visceral metastases in scottish patients with BRCA1/2-defective ovarian cancer: an extension of the ovarian BRCAness phenotype. J Clin Oncol 28 (15): 2505-11, 2010.20406939
Vineyard MA, Daniels MS, Urbauer DL, et al.: Is low-grade serous ovarian cancer part of the tumor spectrum of hereditary breast and ovarian cancer? Gynecol Oncol 120 (2): 229-32, 2011.21126756
Norquist BM, Harrell MI, Brady MF, et al.: Inherited Mutations in Women With Ovarian Carcinoma. JAMA Oncol 2 (4): 482-90, 2016.26720728
Lavie O, Hornreich G, Ben-Arie A, et al.: BRCA germline mutations in Jewish women with uterine serous papillary carcinoma. Gynecol Oncol 92 (2): 521-4, 2004.14766242
Goshen R, Chu W, Elit L, et al.: Is uterine papillary serous adenocarcinoma a manifestation of the hereditary breast-ovarian cancer syndrome? Gynecol Oncol 79 (3): 477-81, 2000.11104623
Beiner ME, Finch A, Rosen B, et al.: The risk of endometrial cancer in women with BRCA1 and BRCA2 mutations. A prospective study. Gynecol Oncol 104 (1): 7-10, 2007.16962648
Segev Y, Iqbal J, Lubinski J, et al.: The incidence of endometrial cancer in women with BRCA1 and BRCA2 mutations: an international prospective cohort study. Gynecol Oncol 130 (1): 127-31, 2013.23562522
Tai YC, Domchek S, Parmigiani G, et al.: Breast cancer risk among male BRCA1 and BRCA2 mutation carriers. J Natl Cancer Inst 99 (23): 1811-4, 2007.18042939
Evans DG, Susnerwala I, Dawson J, et al.: Risk of breast cancer in male BRCA2 carriers. J Med Genet 47 (10): 710-1, 2010.20587410
Warner E, Foulkes W, Goodwin P, et al.: Prevalence and penetrance of BRCA1 and BRCA2 gene mutations in unselected Ashkenazi Jewish women with breast cancer. J Natl Cancer Inst 91 (14): 1241-7, 1999.10413426
Edwards SM, Kote-Jarai Z, Meitz J, et al.: Two percent of men with early-onset prostate cancer harbor germline mutations in the BRCA2 gene. Am J Hum Genet 72 (1): 1-12, 2003.12474142 22375663
Giusti RM, Rutter JL, Duray PH, et al.: A twofold increase in BRCA mutation related prostate cancer among Ashkenazi Israelis is not associated with distinctive histopathology. J Med Genet 40 (10): 787-92, 2003.14569130
Mersch J, Jackson MA, Park M, et al.: Cancers associated with BRCA1 and BRCA2 mutations other than breast and ovarian. Cancer 121 (2): 269-75, 2015.25224030
Mitra A, Fisher C, Foster CS, et al.: Prostate cancer in male BRCA1 and BRCA2 mutation carriers has a more aggressive phenotype. Br J Cancer 98 (2): 502-7, 2008.18182994
Tryggvadóttir L, Vidarsdóttir L, Thorgeirsson T, et al.: Prostate cancer progression and survival in BRCA2 mutation carriers. J Natl Cancer Inst 99 (12): 929-35, 2007.17565157
Agalliu I, Gern R, Leanza S, et al.: Associations of high-grade prostate cancer with BRCA1 and BRCA2 founder mutations. Clin Cancer Res 15 (3): 1112-20, 2009.19188187
Narod SA, Neuhausen S, Vichodez G, et al.: Rapid progression of prostate cancer in men with a BRCA2 mutation. Br J Cancer 99 (2): 371-4, 2008.18577985
Edwards SM, Evans DG, Hope Q, et al.: Prostate cancer in BRCA2 germline mutation carriers is associated with poorer prognosis. Br J Cancer 103 (6): 918-24, 2010.20736950
Gallagher DJ, Gaudet MM, Pal P, et al.: Germline BRCA mutations denote a clinicopathologic subset of prostate cancer. Clin Cancer Res 16 (7): 2115-21, 2010.20215531
Couch FJ, Johnson MR, Rabe KG, et al.: The prevalence of BRCA2 mutations in familial pancreatic cancer. Cancer Epidemiol Biomarkers Prev 16 (2): 342-6, 2007.17301269
Hahn SA, Greenhalf B, Ellis I, et al.: BRCA2 germline mutations in familial pancreatic carcinoma. J Natl Cancer Inst 95 (3): 214-21, 2003.12569143
Murphy KM, Brune KA, Griffin C, et al.: Evaluation of candidate genes MAP2K4, MADH4, ACVR1B, and BRCA2 in familial pancreatic cancer: deleterious BRCA2 mutations in 17%. Cancer Res 62 (13): 3789-93, 2002.12097290
Real FX, Malats N, Lesca G, et al.: Family history of cancer and germline BRCA2 mutations in sporadic exocrine pancreatic cancer. Gut 50 (5): 653-7, 2002.11950811
Dagan E: Predominant Ashkenazi BRCA1/2 mutations in families with pancreatic cancer. Genet Test 12 (2): 267-71, 2008.18439109
Goggins M, Schutte M, Lu J, et al.: Germline BRCA2 gene mutations in patients with apparently sporadic pancreatic carcinomas. Cancer Res 56 (23): 5360-4, 1996.8968085
Lal G, Liu G, Schmocker B, et al.: Inherited predisposition to pancreatic adenocarcinoma: role of family history and germ-line p16, BRCA1, and BRCA2 mutations. Cancer Res 60 (2): 409-16, 2000.10667595
Ozçelik H, Schmocker B, Di Nicola N, et al.: Germline BRCA2 6174delT mutations in Ashkenazi Jewish pancreatic cancer patients. Nat Genet 16 (1): 17-8, 1997.9140390
Ferrone CR, Levine DA, Tang LH, et al.: BRCA germline mutations in Jewish patients with pancreatic adenocarcinoma. J Clin Oncol 27 (3): 433-8, 2009.19064968
National Cancer Institute: DevCan: Probability of Developing or Dying of Cancer Software. Version 6.7.7. Bethesda, Md: Division of Cancer Control & Population Sciences, National Cancer Institute, 2017. Available online with free registration. (https://surveillance.cancer.gov/devcan/download) Last accessed January 18, 2024.
Gumaste PV, Penn LA, Cymerman RM, et al.: Skin cancer risk in BRCA1/2 mutation carriers. Br J Dermatol 172 (6): 1498-506, 2015.25524463
Johansson PA, Nathan V, Bourke LM, et al.: Evaluation of the contribution of germline variants in BRCA1 and BRCA2 to uveal and cutaneous melanoma. Melanoma Res 29 (5): 483-490, 2019.31464824
Anton-Culver H, Cohen PF, Gildea ME, et al.: Characteristics of BRCA1 mutations in a population-based case series of breast and ovarian cancer. Eur J Cancer 36 (10): 1200-8, 2000.10882857
Peelen T, de Leeuw W, van Lent K, et al.: Genetic analysis of a breast-ovarian cancer family, with 7 cases of colorectal cancer linked to BRCA1, fails to support a role for BRCA1 in colorectal tumorigenesis. Int J Cancer 88 (5): 778-82, 2000.11072248
Moslehi R, Chu W, Karlan B, et al.: BRCA1 and BRCA2 mutation analysis of 208 Ashkenazi Jewish women with ovarian cancer. Am J Hum Genet 66 (4): 1259-72, 2000.10739756
Berman DB, Costalas J, Schultz DC, et al.: A common mutation in BRCA2 that predisposes to a variety of cancers is found in both Jewish Ashkenazi and non-Jewish individuals. Cancer Res 56 (15): 3409-14, 1996.8758903
Aretini P, D'Andrea E, Pasini B, et al.: Different expressivity of BRCA1 and BRCA2: analysis of 179 Italian pedigrees with identified mutation. Breast Cancer Res Treat 81 (1): 71-9, 2003.14531499
Kirchhoff T, Satagopan JM, Kauff ND, et al.: Frequency of BRCA1 and BRCA2 mutations in unselected Ashkenazi Jewish patients with colorectal cancer. J Natl Cancer Inst 96 (1): 68-70, 2004.14709740
Niell BL, Rennert G, Bonner JD, et al.: BRCA1 and BRCA2 founder mutations and the risk of colorectal cancer. J Natl Cancer Inst 96 (1): 15-21, 2004.14709734
Chen-Shtoyerman R, Figer A, Fidder HH, et al.: The frequency of the predominant Jewish mutations in BRCA1 and BRCA2 in unselected Ashkenazi colorectal cancer patients. Br J Cancer 84 (4): 475-7, 2001.11207040
Uson PLS, Kunze KL, Golafshar MA, et al.: Germline Cancer Testing in Unselected Patients with Gastric and Esophageal Cancers: A Multi-center Prospective Study. Dig Dis Sci 67 (11): 5107-5115, 2022.35122589
Ku GY, Kemel Y, Maron SB, et al.: Prevalence of Germline Alterations on Targeted Tumor-Normal Sequencing of Esophagogastric Cancer. JAMA Netw Open 4 (7): e2114753, 2021.34251444
Alexandrov LB, Nik-Zainal S, Siu HC, et al.: A mutational signature in gastric cancer suggests therapeutic strategies. Nat Commun 6: 8683, 2015.26511885
Sahasrabudhe R, Lott P, Bohorquez M, et al.: Germline Mutations in PALB2, BRCA1, and RAD51C, Which Regulate DNA Recombination Repair, in Patients With Gastric Cancer. Gastroenterology 152 (5): 983-986.e6, 2017.28024868
Lee YC, Lee YL, Li CY: BRCA Genes and Related Cancers: A Meta-Analysis from Epidemiological Cohort Studies. Medicina (Kaunas) 57 (9): , 2021.34577828
Chenevix-Trench G, Milne RL, Antoniou AC, et al.: An international initiative to identify genetic modifiers of cancer risk in BRCA1 and BRCA2 mutation carriers: the Consortium of Investigators of Modifiers of BRCA1 and BRCA2 (CIMBA). Breast Cancer Res 9 (2): 104, 2007.17466083
Gayther SA, Mangion J, Russell P, et al.: Variation of risks of breast and ovarian cancer associated with different germline mutations of the BRCA2 gene. Nat Genet 15 (1): 103-5, 1997.8988179 97141929
Ford D, Easton DF, Stratton M, et al.: Genetic heterogeneity and penetrance analysis of the BRCA1 and BRCA2 genes in breast cancer families. The Breast Cancer Linkage Consortium. Am J Hum Genet 62 (3): 676-89, 1998.9497246 98163453
Thompson D, Easton D; Breast Cancer Linkage Consortium: Variation in cancer risks, by mutation position, in BRCA2 mutation carriers. Am J Hum Genet 68 (2): 410-9, 2001.11170890 21090506
Thompson D, Easton D; Breast Cancer Linkage Consortium: Variation in BRCA1 cancer risks by mutation position. Cancer Epidemiol Biomarkers Prev 11 (4): 329-36, 2002.11927492 21924588
Scott CL, Jenkins MA, Southey MC, et al.: Average age-specific cumulative risk of breast cancer according to type and site of germline mutations in BRCA1 and BRCA2 estimated from multiple-case breast cancer families attending Australian family cancer clinics. Hum Genet 112 (5-6): 542-51, 2003.12601471
Lubinski J, Phelan CM, Ghadirian P, et al.: Cancer variation associated with the position of the mutation in the BRCA2 gene. Fam Cancer 3 (1): 1-10, 2004.15131399
Satagopan JM, Boyd J, Kauff ND, et al.: Ovarian cancer risk in Ashkenazi Jewish carriers of BRCA1 and BRCA2 mutations. Clin Cancer Res 8 (12): 3776-81, 2002.12473589
Rennert G, Dishon S, Rennert HS, et al.: Differences in the characteristics of families with BRCA1 and BRCA2 mutations in Israel. Eur J Cancer Prev 14 (4): 357-61, 2005.16030426
Rebbeck TR, Mitra N, Wan F, et al.: Association of type and location of BRCA1 and BRCA2 mutations with risk of breast and ovarian cancer. JAMA 313 (13): 1347-61, 2015.25849179
James PA, Sawyer S, Boyle S, et al.: Large genomic rearrangements in the familial breast and ovarian cancer gene BRCA1 are associated with an increased frequency of high risk features. Fam Cancer 14 (2): 287-95, 2015.25678442
Antoniou AC, Pharoah PD, Narod S, et al.: Breast and ovarian cancer risks to carriers of the BRCA1 5382insC and 185delAG and BRCA2 6174delT mutations: a combined analysis of 22 population based studies. J Med Genet 42 (7): 602-3, 2005.15994883
Finkelman BS, Rubinstein WS, Friedman S, et al.: Breast and ovarian cancer risk and risk reduction in Jewish BRCA1/2 mutation carriers. J Clin Oncol 30 (12): 1321-8, 2012.22430266
Rebbeck TR, Friebel TM, Mitra N, et al.: Inheritance of deleterious mutations at both BRCA1 and BRCA2 in an international sample of 32,295 women. Breast Cancer Res 18 (1): 112, 2016.27836010

## Management of Cancer Risks in BRCA1/2 Carriers

Increasing data are available on the outcomes of interventions to reduce risk in people with a genetic susceptibility to breast cancer or ovarian cancer.[1-7] As outlined in other sections of this summary, there is considerable uncertainty regarding the level of cancer risk associated with a positive family history or genetic test. In this setting, personal preferences are likely to be an important factor in patients’ decisions about risk reduction strategies.

### Breast Cancer Screening, Surveillance, and Risk-Reduction Strategies for BRCA1/2 Carriers

#### Screening and surveillance for breast cancer

Refer to the PDQ summary on Breast Cancer Screening for information on screening in the general population.

##### Breast self-examination

In the general population, evidence for the value of breast self-examination (BSE) is limited.

Little direct prospective evidence exists regarding BSE in individuals with an increased risk of breast cancer.[8]

Level of evidence: 5

##### Clinical breast examination (CBE)

Few prospective data exist regarding the utility of CBE in detection of early breast cancer.[8]

Level of evidence: 5

##### Mammography

In the general population, strong evidence suggests that regular mammography screening of women aged 50 to 59 years leads to a 25% to 30% reduction in breast cancer mortality. (Refer to the PDQ summary on Breast Cancer Screening for more information.)

Certain observations raise concerns that carriers of BRCA pathogenic variants may be more prone to radiation-induced breast cancer than women without pathogenic variants. The BRCA1 and BRCA2 proteins are important in cellular mechanisms of DNA damage repair, including those involved in repairing radiation-induced damage. Some studies have suggested intermediate radiation sensitivity in cells that are heterozygous for a BRCA variant, but this is not consistent and varies by experimental system and end point.

Three studies have failed to find convincing evidence of an association between ionizing radiation exposure and increased breast cancer risk in BRCA1 and BRCA2 pathogenic variant carriers.[9 -11] In contrast, two large international studies found evidence of an increased breast cancer risk due to chest x-rays [12] or estimates of total exposure to diagnostic radiation.[13] A large, international, case-control study of 1,601 carriers of pathogenic variants described an increased risk of breast cancer (hazard ratio [HR], 1.54) among women who were ever exposed to chest x-rays, with risk being highest in women aged 40 years and younger, born after 1949, and exposed to x-rays only before age 20 years.[12] Some of the subjects in this study were also included in a larger, more comprehensive analysis of carriers of pathogenic variants from three European centers.[13] In this study of 1,993 carriers of BRCA1 and BRCA2 pathogenic variants from the United Kingdom, France, and the Netherlands, age-specific total diagnostic radiation exposure (e.g., chest x-rays, mammography, fluoroscopy, and computed tomography) estimates were derived from self-reported questionnaires. Women who were exposed to radiation before age 30 years had an increased risk (HR, 1.90; 95% confidence interval [CI], 1.20–3.00) when compared with those who were never exposed. This risk was primarily driven by nonmammographic radiation exposure in women younger than 20 years (HR, 1.62; 95% CI, 1.02–2.58). Subsequently, a prospective study of 1,844 BRCA1 carriers and 502 BRCA2 carriers without a breast cancer diagnosis at study entry, with an average follow-up time of 5.3 years, observed no significant association between prior mammography exposure and breast cancer risk.[11] Additional subgroup analyses in women younger than 30 years demonstrated no association with breast cancer risk.

With the routine use of magnetic resonance imaging (MRI) in carriers of BRCA1 and BRCA2 pathogenic variants, any potential benefit of mammographic screening must be carefully weighed against potential risks, particularly in young women.[14] One study has suggested that the most cost-effective screening strategy in carriers of BRCA1 and BRCA2 pathogenic variants may be annual MRI beginning at age 25 years, with alternating MRI and digital mammography (so that each test is done annually but screening occurs every 6 months) beginning at age 30 years.[15] The National Comprehensive Cancer Network (NCCN) recommends annual breast MRI screening with and without contrast (or mammogram if MRI is unavailable) between the ages of 25 and 29 years in BRCA1/2 carriers. If a breast cancer was diagnosed prior to age 30 years in a patient's relative, individualized breast cancer screening may be warranted. Annual mammogram and breast MRI with and without contrast are recommended between ages 30 and 75 years.[16]

Level of evidence: 2

##### Magnetic resonance imaging

Because of the relative insensitivity of mammography alone in women with inherited breast cancer risk, a number of screening modalities have been investigated in high-risk women, including in BRCA1/2 carriers. Many studies, including relatively large multi-institutional trials, have described breast MRI screening in women at elevated risk for breast cancer.[17-19]

Despite some limitations, these studies consistently demonstrate that breast MRI is more sensitive than mammography or ultrasound at detecting breast cancer in high-risk women.[17,18,20-23] Most cancers in these programs were detected via screening, with only 6% of cancers presenting in the interval between screenings. The sensitivity of MRI (as defined by the study methodology) ranged from 71% to 100%. In the combined studies, 77% of cancers were identified by MRI, and 42% were identified by mammography.

However, breast MRI may have reduced specificity when compared with other breast cancer screening methods.[20,21] For example, in one study, 16.5% of participants were recalled for additional screening after receiving breast MRI, and 11% of the first-round biopsies in this group were benign.[20] These rates declined significantly during later screening rounds. The benign biopsy rates were 6.6% in the second round and 4.7% in the third round. In a second study, Magnetic Resonance Imaging for Breast Screening (MARIBS), the recall rate was 10.7% per year.[21] The aggregate surgical biopsy rate was 9 per 1,000 screening episodes, though this figure may underestimate the burden because follow-up ultrasounds, core-needle biopsies, and fine-needle aspirations were not included in the numerator of the MARIBS calculation.[21] The positive predictive value (PPV) of MRI has been calculated differently in various series and fluctuates somewhat, depending on whether all abnormal examinations or only examinations that result in a biopsy are counted in the denominator. Generally, the PPV of a recommendation for tissue sampling (as opposed to further investigation) is in the range of 50% in most series.

A systematic review has also shown that breast MRI is better at detecting breast cancer than mammography alone in young women with high breast cancer risk. However, mammogram may detect some lesions (i.e., DCIS) that are not easily identified by MRI.[24 ,25] In turn, the American Cancer Society and NCCN have recommended annual breast MRI screening with and without contrast starting at age 25 years and annual mammogram screening starting at age 30 years for women who are BRCA1 or BRCA2 carriers. If a breast cancer was diagnosed prior to age 30 years in a patient's relative, individualized MRI screening may be warranted.[16,26]

Despite the apparent sensitivity of MRI screening, some women screened with MRI will develop life-threatening breast cancer. In a prospective study of 51 carriers of BRCA1 pathogenic variants and 41 carriers of BRCA2 pathogenic variants screened with annual mammograms and MRIs, 11 breast cancers (9 invasive and 2 DCIS) were detected. Six cancers were first detected on MRI, three were first detected by mammogram, and two were interval cancers. All breast cancers occurred in carriers of BRCA1 pathogenic variants, suggesting a continued high risk of BRCA1-related breast cancer after oophorectomy in the short term. These results suggest that surveillance and prevention strategies may have differing outcomes in carriers of BRCA1 and BRCA2 pathogenic variants.[27]

It is unclear whether mammography and MRI should be done simultaneously or in an alternating fashion (each test is done annually but screening occurs every 6 months). One study has suggested that the most cost-effective screening strategy in carriers of BRCA1 and BRCA2 pathogenic variants may be annual MRI beginning at age 25 years, with alternating MRI and digital mammography beginning at age 30 years.[15]

Evidence does not support the use of routine MRI after risk-reducing mastectomy (RRM). A retrospective review of 159 women (including 58 BRCA1/2 carriers) who underwent RRM reported a low yield of breast cancers detected by annual MRI screening over an 8-year period. MRI was negative in 98% of patients and was associated with a false-positive rate of 90%.[28]

In summary, evidence strongly supports the integral role of breast MRI in breast cancer surveillance for carriers of BRCA1/BRCA2 pathogenic variants.

Level of evidence: 3

##### Ultrasound

Several studies have reported instances of breast cancer detected by ultrasound that were missed by mammography, as discussed in one review.[29] However, ultrasound screening increases false-positive rates and appears to have a limited benefit in combination with MRI. In a multicenter study of 171 women (92% of whom were carriers of BRCA1/BRCA2 pathogenic variants) undergoing simultaneous mammography, MRI, and ultrasound, no cancers were detected by ultrasound alone.[30] Uncertainties about ultrasound include the effect of screening on mortality, the rate and outcome of false-positive results, and access to experienced breast ultrasonographers.

Level of evidence: 3

#### Breast cancer screening in individuals diagnosed with ovarian cancer

Mathematical modeling suggests that for women with BRCA-associated ovarian cancers, breast cancer screening should consist of mammography and CBE. The consideration of MRI and/or risk-reducing mastectomy may be beneficial for women with early-stage ovarian cancers or for long-term ovarian cancer survivors.[31]

#### Risk-reducing strategies for breast cancer

##### Risk-reducing mastectomy (RRM) for unaffected females

Because there are no randomized, prospective trials of RRM versus observation, data are limited to cohort and case-control studies. The available data demonstrate that RRM does decrease breast cancer incidence in high-risk patients,[32-34] but overall survival (OS) correlates more closely with the overall risk from the primary incidence of breast cancer.

The Prevention and Observation of Surgical Endpoints study group also estimated the degree of breast cancer risk reduction after RRM in carriers of BRCA1/BRCA2 pathogenic variants. The rate of breast cancer in 105 carriers of pathogenic variants who underwent bilateral RRM was compared with that of 378 carriers who did not choose surgery. Bilateral mastectomy reduced the risk of breast cancer by approximately 90% after a mean follow-up period of 6.4 years.[3]

A computer-simulated survival analysis using a Monte Carlo model included breast MRI, mammography, RRM, and risk-reducing salpingo-oophorectomy (RRSO) and examined the impact of each intervention separately on carriers of BRCA1 and BRCA2 pathogenic variants.[5] The most effective strategy was RRSO at age 40 years and RRM at age 25 years, with survival at age 70 years approaching that of the general population. However, delaying mastectomy until age 40 years, or substituting RRM with breast MRI and mammography screening, had little impact on survival estimates. For example, replacing RRM with MRI-based screening in women with RRSO at age 40 years led to a 3% to 5% decrement in survival compared with RRM at age 25 years.[35] As with any models, numerous assumptions cause uncertainty. However, these studies provide additional information for women and their providers who are making these difficult decisions.

Level of evidence: 3ai

##### RRM for affected females

If RRM is effective at lowering breast cancer risk in unaffected women, what is its role in women with unilateral breast cancer? This question often arises in discussions about surgical options with women who have unilateral breast cancer and hereditary risks. This section addresses the role of contralateral risk-reducing mastectomy (CRRM) in women being treated with mastectomy. When the appropriateness of CRRM is being assessed for women with unilateral breast cancer, the first task is to determine the risk of contralateral breast cancer (CBC).

In carriers of BRCA pathogenic variants with a diagnosis of breast cancer, the risk of a second, unrelated breast cancer is related to age at initial diagnosis, biology, and systemic therapies used, but is clearly higher than that in the general population (approximately 0.3% per year in the general population).[36,37] (Refer to the Contralateral breast cancer (CBC) risk section of this summary for more information about CBC risk in individuals with BRCA pathogenic variants.) In carriers of BRCA pathogenic variants whose first cancer has an excellent prognosis, estimating the risk of a second, unrelated breast cancer is important for informing their decision to undergo risk-reducing surgery and has been described in this setting to improve survival.[38] The timing of genetic testing and knowledge of BRCA pathogenic variant status may influence surgical decision making, may prevent subsequent surgeries, and may influence follow-up care. Therefore, for individuals at increased risk of carrying a BRCA pathogenic variant, it is important that genetic testing be considered in advance of surgery, when possible.[39]

A retrospective study of 593 carriers of BRCA1 and BRCA2 pathogenic variants included 105 women with unilateral breast cancer who underwent CRRM and had a 10-year survival rate of 89%, compared with 71% in the group that did not undergo contralateral risk-reducing surgery (P < .001).[4] This study was limited by several factors, such as the lack of information regarding breast cancer screening, grade, and estrogen receptor (ER) status in a large portion of this sample.

A Dutch cohort of 583 patients identified between 1980 and 2011, who had both a BRCA pathogenic variant and a diagnosis of unilateral breast cancer, were evaluated for the effect of CRRM.[40] With a median follow-up period of 11.4 years, 242 of the patients (42%) underwent RRM (193 carriers of BRCA1 pathogenic variants and 49 carriers of BRCA2 pathogenic variants) at differing times after their diagnoses. Improved OS was observed in the RRM group when compared with the surveillance group (HR, 0.49; 95% CI, 0.29–0.82), with improvements most pronounced in those diagnosed before age 40 years, with low tumor grades, and non–triple-negative subtypes. In an attempt to control for the bias of time to surgery, the authors included a separate evaluation of women who were known to be disease free 2 years after the primary cancer diagnosis (HR, 0.55; 95% CI, 0.32–0.95). Additionally, the group who underwent RRM was more likely to undergo bilateral salpingo-oophorectomy and systemic chemotherapy, which may influence the significance of these survival findings.

A retrospective study of 390 women with early-stage breast cancer who were from families with a known BRCA1/BRCA2 pathogenic variant found a significant improvement in survival for women who underwent RRM when compared with those who chose unilateral mastectomy.[38] Patients were followed for a median of 14.3 years (range, 0.1–20.0 y). A multivariate analysis controlling for age at diagnosis, year of diagnosis, treatment, and other prognostic factors found that CRRM was associated with a 48% reduction in death from breast cancer. This was a relatively small study, and although the authors adjusted for multiple factors, residual confounding factors may have influenced the results.

All of these studies are limited by the biases introduced in relatively small, retrospective studies among very select populations. There is often limited data on potential confounding variables such as socioeconomic status, comorbidities, and access to care. It has been suggested that women who elect to undergo RRM are healthier by virtue of being able to tolerate more extensive surgery. This theory is supported by one study that used Surveillance, Epidemiology, and End Results (SEER) Program data to examine the association between CRRM and outcomes among women with unilateral breast cancer stages I through III. Results showed a reduction in all-cause mortality and breast cancer–specific mortality, and also in noncancer event mortality, a finding that would not be expected to be related to CRRM.[41]

Level of evidence: 3ai

##### Nipple-sparing mastectomy

The option of nipple-sparing mastectomy (NSM) in carriers of BRCA pathogenic variants undergoing risk-reducing procedures has been controversial because of concerns about increased breast tissue left behind at surgery to keep the nipple-areolar complex (NAC) viable. The ability to leave behind minimal residual tissue, however, may be related to experience and technique. In a retrospective review of NSM performed in carriers of BRCA pathogenic variants at two hospitals between 2007 and 2014, NSM was performed on 397 breasts in 201 carriers of BRCA pathogenic variants.[42] This study included both unaffected and affected women. Incidental cancers were found in 4 of 150 RRM patients (2.7%) and 2 of 51 cancer patients (3.9%). With a mean follow-up period of 32.6 months (range, 1.0–76.0 months), there were four subsequent cancer events that included two patients with axillary recurrences, one patient with a local and distant recurrence 11 months after her original NSM, and one patient who developed a new cancer in the inferior portion of her breast, with no recurrences at the NAC. A study of 177 NSMs performed in 89 carriers of BRCA pathogenic variants between 2005 and 2013 reported similar, excellent local control rates. Sixty-three patients had risk-reducing NSM (median follow-up period, 26 months; range, 11–42 months), and 26 patients had NSM and a diagnosis of breast cancer (median follow-up period, 28 months; range, 15–43 months). Five patients required further nipple excision. There were no local recurrences or newly diagnosed breast cancers.[43] Although the median follow-up time was short (34 months), NSM appeared to be a safe alternative to traditional mastectomy in appropriately selected patients with BRCA pathogenic variants.[44]

Level of evidence: 3aii

##### Incidence of breast cancer or other lesions in RRM

The predominant histopathological findings at the time of RRM in unaffected women with pathogenic BRCA variants are proliferative lesions that do not require additional treatment. Studies describing histopathological findings in RRM specimens from women with BRCA1 or BRCA2 pathogenic variants have been somewhat inconsistent. In two series, proliferative lesions associated with an increased risk of breast cancer (lobular carcinoma in situ, atypical lobular hyperplasia, atypical ductal hyperplasia, and DCIS) were noted in 37% to 46% of women with pathogenic variants who underwent either unilateral or bilateral RRM.[45-47] In these series, 13% to 15% of patients were found to have previously unsuspected DCIS in the prophylactically removed breast. Among 47 cases of RRM or contralateral mastectomies performed in known carriers of BRCA1 or BRCA2 pathogenic variants from Australia, three (6%) cancers were detected at the time of surgery.[48] In general, histopathologic findings in RRM specimens do not impact management.

##### Risk-reducing salpingo-oophorectomy (RRSO) for breast cancer risk reduction

In the general population, removal of both ovaries has been associated with a reduction in breast cancer risk of up to 75%, depending on parity, weight, and age at time of artificial menopause. (Refer to the PDQ summary on Breast Cancer Prevention for more information.) A Mayo Clinic study of 680 women at various levels of familial risk found that in women younger than 60 years who had bilateral oophorectomy, the likelihood of breast cancers developing was reduced for all risk groups.[49]

Evidence regarding the effect of RRSO on breast cancer risk has evolved. Early small studies suggested RRSO provided a protective benefit against developing breast cancer. A meta-analysis of RRSO and breast and ovarian/fallopian tube cancers in carriers of BRCA1/BRCA2 pathogenic variants reported that RRSO was associated with a significant reduction in breast cancer risk (overall: HR, 0.49; 95% CI, 0.37–0.65; BRCA1: HR, 0.47; 95% CI, 0.35–0.64; BRCA2: HR, 0.47; 95% CI, 0.26–0.84).[50] However, a cohort study of 822 BRCA1/BRCA2 pathogenic variant carriers conducted in the Netherlands (where carrier screening is performed nationwide) did not observe a reduction in breast cancer risk after RRSO (HR, 1.09; 95% CI, 0.67–1.77).[51] The authors presented evidence of methodological biases from earlier studies regarding RRSO and breast cancer risk. Discussion of this bias has led to additional reanalyses of data [52] and new studies, some of which support a decreased association in breast cancer from RRSO.[53,54] Other cohort studies have not found an association between RRSO and breast cancer risk.[55]

A prospective, multicenter, cohort study of 2,482 carriers of BRCA1/BRCA2 pathogenic variants reported an association between RRSO and a reduction in all-cause mortality (HR, 0.40; 95% CI, 0.26–0.61), breast cancer–specific mortality (HR, 0.44; 95% CI, 0.26–0.76), and ovarian cancer–specific mortality (HR, 0.21; 95% CI, 0.06–0.80).[2] A subsequent meta-analysis confirmed the impact of RRSO on all-cause mortality (HR, 0.32; 95% CI, 0.27–0.38) in carriers of BRCA1 and BRCA2 pathogenic variants, including those with and without a personal histories of breast cancer.[56]

For more information, see the Hormone Replacement Therapy in Carriers of BRCA1/2 Pathogenic Variants section.

Level of evidence: 3ai

##### Chemopreventive agents for reducing breast cancer risk

Tamoxifen (a synthetic antiestrogen) increases breast-cell growth inhibitory factors and concomitantly reduces breast-cell growth stimulatory factors. The National Surgical Adjuvant Breast and Bowel Project Breast Cancer Prevention Trial (NSABP-P-1), a prospective, randomized, double-blind trial, compared tamoxifen (20 mg/day) with placebo for 5 years in high-risk women (defined by a Gail model risk score >1.66, age >60 y, or lobular carcinoma in situ). Tamoxifen was shown to reduce the risk of invasive breast cancer by 49%. The protective effect was largely confined to ER-positive breast cancer, which was reduced by 69%. The incidence of ER-negative cancer was not significantly reduced.[57] Similar reductions were noted in the risk of preinvasive breast cancer. Reductions in breast cancer risk were noted both among women with a family history of breast cancer and among those without a family history. An increased incidence of endometrial cancers and thrombotic events occurred among women older than 50 years. Interim data from two European tamoxifen prevention trials did not show a reduction in breast cancer risk with tamoxifen after a median follow-up of 48 months [58] or 70 months,[59] respectively. In one trial, however, reduction in breast cancer risk was seen among a subgroup who also used hormone replacement therapy (HRT).[58] These trials varied considerably in study design and populations. (Refer to the PDQ summary on Breast Cancer Prevention for more information.)

Subsequently, the International Breast Cancer Intervention Study 1 (IBIS-1) breast cancer prevention trial randomly assigned 7,154 women between the ages of 35 and 70 years to receive tamoxifen or placebo for 5 years. Eligibility for the trial was based on family history or abnormal benign breast disease. At a median follow-up of 16 years, there was a 29% reduction in risk of breast cancer in the tamoxifen arm (HR, 0.71; 95% CI, 0.60–0.83). There was a 43% reduction in risk for invasive ER-positive breast cancer (HR, 0.66; 95% CI, 0.54–0.81) and a 35% reduction in risk for DCIS (HR, 0.65; 95% CI 0.43–1.00). There was no reduction in risk of invasive ER-negative breast cancer.[60] These findings confirm those of the Breast Cancer Prevention Trial (P-1).[57]

Level of evidence (tamoxifen in a high-risk population): 1aii

A substudy of the NSABP-P-1 trial evaluated the effectiveness of tamoxifen in preventing breast cancer in carriers of BRCA1/BRCA2 pathogenic variants older than 35 years. BRCA2-positive women benefited from tamoxifen to the same extent as BRCA1/BRCA2 pathogenic variant–negative participants; however, tamoxifen use among healthy women with BRCA1 pathogenic variants did not appear to reduce breast cancer incidence. These data must be viewed with caution because of the small number of carriers of pathogenic variants in the sample (8 BRCA1 carriers and 11 BRCA2 carriers).[61]

Level of evidence: 1aii

In contrast to the very limited data on primary prevention in carriers of BRCA1 and BRCA2 pathogenic variants with tamoxifen, several studies have found a protective effect of tamoxifen on the risk of CBC.[62-64] In one study involving approximately 600 carriers of BRCA1/BRCA2 pathogenic variants, tamoxifen use was associated with a 51% reduction in CBC.[62] An update to this report examined 285 carriers of BRCA1/BRCA2 pathogenic variants with bilateral breast cancer and 751 carriers of BRCA1/BRCA2 pathogenic variants with unilateral breast cancer (40% of these patients were included in their initial study). Tamoxifen was associated with a 50% reduction in CBC risk in carriers of BRCA1 pathogenic variants and a 58% reduction in carriers of BRCA2 pathogenic variants. Tamoxifen did not appear to confer benefit in women who had undergone an oophorectomy, although the numbers in this subgroup were quite small.[64] Another study that involved 160 carriers of BRCA1/BRCA2 pathogenic variants demonstrated that tamoxifen use after the treatment of breast cancer with lumpectomy and radiation was associated with a 69% reduction in the risk of CBC.[63] In another study, 2,464 carriers of BRCA1/BRCA2 pathogenic variants with a personal history of breast cancer were identified from three family cohorts. Using both retrospective and prospective data, researchers found a significant decrease in the risk of CBC among women who received adjuvant tamoxifen therapy after their diagnosis. This association persisted after researchers adjusted for age at diagnosis and the ER status of the first cancer. A major limitation of this study is the lack of information on ER status of the first breast cancer in 56% of the women.[65] These studies are limited by their retrospective, case-control designs and the absence of information regarding ER status in the primary tumor.

The STAR trial (https://www.cancer.gov/clinicaltrials/NCT00003906) (NSABP-P-2) included more than 19,000 women and compared 5 years of raloxifene versus tamoxifen in reducing the risk of invasive breast cancer.[66] There was no difference in incidence of invasive breast cancer at a mean follow-up period of 3.9 years. However, there were fewer noninvasive cancers in the tamoxifen group. The incidence of thromboembolic events and hysterectomy was significantly lower in the raloxifene group. Detailed quality-of-life (QOL) data demonstrate slight differences between the two arms.[67] Data regarding efficacy in carriers of BRCA1 or BRCA2 pathogenic variants are not available. (Refer to the PDQ summary on Breast Cancer Prevention for more information about the use of selective ER modulators and aromatase inhibitors in the general population, including postmenopausal women.)

Another case-control study of carriers of pathogenic variants and noncarriers identified through ascertainment of women with bilateral breast cancer found that systemic adjuvant chemotherapy reduced CBC risk among carriers of pathogenic variants (RR, 0.5; 95% CI, 0.2–1.0). Tamoxifen was associated with a nonsignificant risk reduction (RR, 0.7; 95% CI, 0.3–1.8). Similar risk reduction was seen in noncarriers. However, given the higher absolute CBC risk in carriers, there is potentially a greater impact of adjuvant treatment in risk reduction.[68]

The effect of tamoxifen on ovarian cancer risk was studied in 714 carriers of BRCA1 pathogenic variants. All subjects had a prior histories of breast cancer. Use of tamoxifen was not associated with an increased risk of subsequent ovarian cancers (odds ratio [OR], 0.78; 95% CI, 0.46–1.33).[69]

### Ovarian Cancer Screening, Surveillance, and Risk-Reduction Strategies for BRCA1/2 Carriers

#### Risk-reducing strategies for ovarian cancer

##### Risk-reducing salpingo-oophorectomy for ovarian cancer risk reduction

RRSO in BRCA1/2 carriers is an effective strategy to reduce the risk of ovarian and tubal cancers. Numerous studies have found that women with an inherited risk of breast and ovarian cancer have a decreased risk of ovarian cancer after RRSO. (Refer to the RRSO for breast cancer risk reduction section for more information on RRSO's effect on breast cancer risk.) A prospective, single-institution study of 170 women with BRCA1 or BRCA2 pathogenic variants showed the HR was 0.15 (95% CI, 0.02–1.31) for ovarian, fallopian tube, or primary peritoneal cancers. The HR was 0.32 (95% CI, 0.08–1.2) for breast cancers after bilateral salpingo-oophorectomy.[70] The HR for either cancer was 0.25 (95% CI, 0.08–0.74). A prospective multicenter study of 1,079 women who were followed up for a median period of 30 to 35 months found that RRSO is highly effective in reducing ovarian cancer risk in carriers of BRCA1 and BRCA2 pathogenic variants. This study also showed that RRSO was associated with reductions in breast cancer risk in both carriers of BRCA1 and BRCA2 pathogenic variants. However, the breast cancer risk reduction was more pronounced in BRCA2 carriers (HR, 0.28; 95% CI, 0.08–0.92).[6] A meta-analysis of all reports of RRSO and breast and ovarian/fallopian tube cancers in carriers of BRCA1/BRCA2 pathogenic variants confirmed that RRSO was associated with a significant reduction in risk of ovarian or fallopian tube cancers (HR, 0.21; 95% CI, 0.12–0.39). The study also found a significant reduction in risk of breast cancer (overall: HR, 0.49; 95% CI, 0.37–0.65; BRCA1: HR, 0.47; 95% CI, 0.35–0.64; BRCA2: HR, 0.47; 95% CI, 0.26–0.84).[50] Subsequently, a matched case-control study of 2,854 pairs of women with a BRCA1 or BRCA2 pathogenic variant with or without breast cancer showed a greater breast cancer risk reduction with surgical menopause (OR, 0.52; 95% CI, 0.40–0.66) than with natural menopause (OR, 0.81; 95% CI, 0.62–1.07). This study also reported a highly significant reduction in breast cancer risk among women who had an oophorectomy after natural menopause (OR, 0.13; 95% CI, 0.02–0.54; P = .006).[71] Another study of 5,783 women with BRCA1 or BRCA2 pathogenic variants who were followed up for an average of 5.6 years reported that 68 of 186 women who developed either ovarian, fallopian, or peritoneal cancers had died. The HR for these cancers with bilateral oophorectomy was 0.20 (95% CI, 0.13–0.30; P = .001). In carriers of BRCA pathogenic variants without a history of cancer, the HR for all-cause mortality to age 70 years associated with oophorectomy was 0.23 (95% CI, 0.13–0.39; P < .001).[7]

In addition to a reduction in risk of ovarian and breast cancer, RRSO may also significantly improve OS and breast and ovarian cancer–specific survival. A prospective cohort study of 666 women with germline pathogenic variants in BRCA1 and BRCA2 found an HR for overall mortality of 0.24 (95% CI, 0.08–0.71) in women who had RRSO compared with women who did not.[72] This study provides the first evidence to suggest a survival advantage among women undergoing RRSO.

Level of evidence: 2aii

###### Occult cancers and premalignant lesions found during RRSO

Studies on the associations between RRSO and cancer risk reduction have begun to clarify the spectrum of occult cancers that can be discovered at the time of surgery. Primary fallopian tube cancers, primary peritoneal cancers, and occult ovarian cancers have all been reported. Several case series have reported on the prevalence of malignant findings in pathogenic variant carriers undergoing risk-reducing oophorectomies. In studies with 50 or more subjects, prevalence of malignant findings ranged from 1.2% to 11%.[70,73-82] In the Gynecologic Oncology Group (GOG)–199 study of 966 women who were at high risk of ovarian cancer, the incidence of occult cancers was highest in BRCA1 carriers (4.6%), followed by BRCA2 carriers (3.5%), and noncarriers (0.5%).[83] The odds of an occult pathological finding was also four times higher in postmenopausal women. Performing RRSOs at specialty gynecologic cancer centers may decrease risk for subsequent primary peritoneal cancers. A study from the United Kingdom found an occult cancer rate of 2.4% and a HR of 0.03 for peritoneal cancers (95% CI, 0.001–0.13) when surgery was performed at a specialty center.[84] In contrast, the HR for peritoneal cancers was 0.11 (95% CI, 0.02–0.37) when surgery was performed at a nonspecialty center.

In addition to occult cancers, premalignant lesions have also been described in fallopian tube tissue removed during RRSO. These pathological findings were consistent with the identification of germline BRCA1 and BRCA2 pathogenic variants in women affected with both fallopian tube and primary peritoneal cancers.[77,85-90] In a series of 12 women with BRCA1 pathogenic variants undergoing risk-reducing surgeries, 11 had hyperplastic or dysplastic lesions identified in the epithelium of the fallopian tubes.[91] Lesions were multifocal in several cases. One study suggested that there was a causal relationship between early/intraepithelial fallopian tube carcinomas and subsequent invasive serous carcinomas of the fallopian tubes, ovaries, or peritoneum.[92] For more information, see the Pathologies of BRCA1/2-associated ovarian, fallopian tube, and primary peritoneal cancers section.

Evidence shows that RRSO best practices include routine collection of peritoneal washings and careful adherence to comprehensive pathological evaluation of the entire adnexa with the use of serial sectioning.[79,93,94]

The peritoneum appears to remain at low risk for Müllerian-type adenocarcinoma, even after RRSO.[95] Of the 324 women from the Gilda Radner Familial Ovarian Cancer Registry who underwent risk-reducing oophorectomies, six (1.8%) subsequently developed primary peritoneal carcinomas.[96] A follow-up period was not specified in this study. A total of 238 individuals in the Creighton Registry with BRCA1/BRCA2 pathogenic variants underwent risk-reducing oophorectomies.[97] Five of these individuals (2.1%) subsequently developed intra-abdominal carcinomatosis. Notably, all five of them had BRCA1 pathogenic variants. A study of 1,828 women with a BRCA1 or BRCA2 pathogenic variant found that they had a 4.3% risk of developing primary peritoneal cancer 20 years after undergoing RRSO.[98]

###### Outcomes of occult lesions after RRSO

There are limited data regarding outcomes of BRCA1 and BRCA2 carriers with occult lesions found during RRSO. In a multi-institution study of 32 women with invasive carcinomas (n = 15) or serous tubal intraepithelial carcinomas (STIC) (n = 17), 47% of women with invasive cancer had a recurrence at a median time of 32.5 months after RRSO, with an OS rate of 73%.[99] A subsequent single-institution study of 26 occult, invasive ovarian carcinomas found that 31% of patients had stage I disease after surgical staging.[100] None of these patients had recurrent disease after a median follow-up period of 67.3 months.

Another study confirmed the malignant potential of STIC lesions. While 3 of 243 women (1.2%) with benign pathology found during RRSO subsequently developed primary peritoneal carcinomas, 2 of 9 women (22%) with STIC lesions developed high-grade, serous pelvic carcinomas after a median follow-up time of 63 months.[101] Of the women with intraepithelial lesions, one patient (approximately 6%) had a recurrence after 43 months, suggesting that these two entities have different disease processes. The largest series of STIC lesions was collected in a meta-analysis of 17 RRSO studies that included individual data on 115 patients. This study found that the HR for developing peritoneal carcinomas was 33.9 (95% CI, 15.6–73.9).[95] The 5- and 10-year risks of peritoneal carcinoma after developing a STIC lesion were 10.5% and 27.5%, respectively. The 5- and 10-year risks of peritoneal carcinoma when participants did not have a STIC lesion were 0.3% and 0.9%, respectively.

###### Timing of RRSO

Given current ovarian cancer screening limitations and the high risk of disease associated with BRCA1 and BRCA2 pathogenic variants, NCCN guidelines recommend RRSO as an effective risk-reducing option. Ovarian cancer onset typically occurs 8 to 10 years later in patients with a BRCA2 pathogenic variant than in patients with a BRCA1 pathogenic variant. Hence, NCCN states that it is reasonable to postpone RRSO until age 40 to 45 years in most patients with a BRCA2 pathogenic variant. However, RRSO may be performed at a younger age if individuals with a BRCA2 pathogenic variant have a family member who had ovarian cancer at a young age.[102] Optimal timing for RRSO is individualized, but evaluating a woman's risk of ovarian cancer based on pathogenic variant status can be helpful in the decision-making process. In a large study of American BRCA1 and BRCA2 families, age-specific cumulative risk of ovarian cancer at age 40 years was 4.7% for BRCA1 carriers and 1.9% for BRCA2 carriers.[103] In a combined analysis of 22 studies of BRCA1 and BRCA2 carriers, risk of ovarian cancer for BRCA1 carriers increased the most from the ages of 40 to 50 years. The risk of ovarian cancer for BRCA2 carriers increased sharply from the ages of 50 to 60 years.[104] A Markov model studying a hypothetical cohort of patients with BRCA1/BRCA2 pathogenic variants found that the optimal strategy for improving survival was to proceed with RRSO as early as possible.[105] However, this mathematical model did not consider patient decision making. In this model, the ovarian cancer cluster region may be associated with lower life expectancy estimates when compared with the breast cancer cluster regions or the noncluster regions. However, this did not significantly change life expectancy outcomes unless RRSO was significantly delayed. In summary, women with BRCA1 pathogenic variants may want to consider RRSO for ovarian cancer risk reduction at an earlier age than women with BRCA2 pathogenic variants.

###### Concomitant hysterectomy at time of RRSO

The role of concomitant hysterectomy at the time of RRSO in BRCA1/BRCA2 carriers is controversial. Some reports have suggested an increased incidence of uterine carcinoma in BRCA1/BRCA2 carriers,[106] whereas others have not confirmed an elevated risk of serous uterine cancer.[107] A prospective study of 857 women suggested that an increased incidence of uterine cancer occurred in BRCA1 carriers who used tamoxifen.[108] The same research group confirmed this finding in a later study of 4,456 BRCA1/BRCA2 carriers.[109] Even with tamoxifen use, the excess risk of endometrial cancer was small, with a 10-year cumulative risk of 2%.[109] In addition, the use of tamoxifen can now be minimized, given the options of raloxifene (which does not increase the risk of uterine cancer) and aromatase inhibitors for breast cancer prevention in postmenopausal women. Concomitant hysterectomy can simplify the hormone replacement regimen for BRCA1/BRCA2 carriers who take hormones. After hysterectomy, women can take estrogen alone (which does not increase the risk of breast cancer), without progestins, eliminating the risk of endometrial pathology. For more information, see the HRT in Carriers of BRCA1/2 Pathogenic Variants section.

Studies have shown that removing the uterus is not necessary to reduce cancer risk. BRCA1/BRCA2 pathogenic variant prevalence was not increased in 200 Ashkenazi Jewish women with endometrial carcinomas or in 56 unselected women with uterine papillary serous carcinomas.[107,110] The cumulative risk of endometrial cancer in BRCA1/BRCA2 carriers with ER-positive breast cancer (all treated with tamoxifen) may be one factor to consider when counseling this population about risk-reducing hysterectomy.[108,111] Hysterectomy may also be considered in young, unaffected BRCA1/BRCA2 carriers who may desire HRT but for whom hysterectomy would offer a simplified hormone regimen (i.e., given estrogen only). In addition, aggregate data suggest that risk from residual fallopian tube tissue after RRSO is the least compelling reason to suggest hysterectomy.

###### Morbidity, mortality, and quality of life (QOL) considerations after RRSO

For more information, see the Psychosocial outcomes associated with RRSO section in Genetics of Breast and Gynecologic Cancers.

For women who are premenopausal at the time of RRSO, the symptoms of surgical menopause (e.g., hot flashes, mood swings, weight gain, and genitourinary complaints) can cause a significant impairment in their QOL. To reduce the impact of these symptoms, providers often prescribe a time-limited course of systemic HRT after surgery. In one longitudinal cohort, 61% of patients (mean age, 42 y) reported using HRT after having RRSO.[112] Factors associated with the use of HRT included young age at surgery, a high level of education, and RRM. For more information, see the HRT in Carriers of BRCA1/2 Pathogenic Variants section.

Studies have examined the effect of RRSO on QOL. One study examined 846 high-risk women, of whom 44% underwent RRSO and 56% participated in periodic screening.[113] Of the 368 BRCA1/BRCA2 carriers, 72% underwent RRSO. No significant differences were observed in QOL scores (as assessed by the Short Form-36) between those who underwent RRSO, those who underwent screening, or those in the general population. However, women who underwent RRSO had fewer breast and ovarian cancer worries (P < .001) and more favorable cancer risk perception (P < .05). These individuals also had more endocrine symptoms (P < .001) and decreased sexual functioning (P < .05). Of note, 37% of women used HRT after RRSO, although 62% were either perimenopausal or postmenopausal.[113] Researchers then examined 450 premenopausal high-risk women who had chosen either RRSO (36%) or screening (64%). Forty-seven percent of individuals in the RRSO group used HRT. HRT users (n = 77) had fewer vasomotor symptoms than nonusers (n = 87; P < .05), but they had more vasomotor symptoms than women in the screening group (n = 286). Likewise, women who underwent RRSO and used HRT had more sexual discomfort due to vaginal dryness and dyspareunia than those in the screening group (P < .01). While such symptoms improved with HRT use, HRT was not completely effective. Additional research is warranted to address these important issues.

The long-term nononcologic effects of RRSO in BRCA1/BRCA2 carriers are unknown. In the general population, RRSO has been associated with increased risks of cardiovascular disease, dementia, death from lung cancer, and overall mortality.[114-118] When age at oophorectomy was analyzed, the most detrimental effects were seen in women who underwent RRSO before age 45 years and did not take estrogen replacement therapy.[114] In addition, BRCA1/BRCA2 carriers who undergo RRSO may have increased risk of metabolic syndrome.[119] RRSO has also been associated with an improvement in short-term mortality in this population.[72] The benefits related to cancer risk reduction after RRSO are clear, but further data are needed on the long-term nononcologic risks and benefits.

##### Chemopreventive agents for reducing ovarian cancer risk

Oral contraceptives (OCs) have been shown to have a protective effect against ovarian cancer in the general population.[120] Several studies, including a large, multicenter, case-control study, showed a protective effect,[121-125] while one population-based study from Israel failed to demonstrate a protective effect.[126]

There has been great interest in determining whether a similar benefit extends to women who are at increased genetic risk of ovarian cancer. A multicenter study of 799 ovarian cancer patients with BRCA1 or BRCA2 pathogenic variants, and 2,424 control patients without ovarian cancer but with a BRCA1 or BRCA2 pathogenic variant, showed a significant reduction in ovarian cancer risk with use of OCs (OR, 0.56; 95% CI, 0.45–0.71). Compared with never-use of OCs, duration up to 1 year was associated with an OR of 0.67 (95% CI, 0.50–0.89). The OR for each year of OC use was 0.95 (95% CI, 0.92–0.97), with a maximum observed protection at 3 years to 5 years of use.[125] This study included women from a prior study by the same authors and confirmed the results of that prior study.[121] A population-based case-control study of ovarian cancer did not find a protective benefit of OC use in carriers of BRCA1 or BRCA2 pathogenic variants (OR, 1.07 for ≥5 years of use), although they were protective, as expected, among noncarriers (OR, 0.53 for ≥5 years of use).[126] A small, population-based, case-control study of 36 carriers of BRCA1 pathogenic variants, however, observed a similar protective effect in both carriers of pathogenic variants and noncarriers (OR, approximately 0.5).[124] A larger case-control study of women with pathogenic variants in BRCA1 demonstrated maximum benefit after 5 years of OC use, while women with pathogenic variants in BRCA2 seemed to reach maximum benefit after 3 years of OC use.[127] A multicenter study of subjects drawn from numerous registries observed a protective effect of OCs among the 147 carriers of BRCA1 or BRCA2 pathogenic variants, with ovarian cancer compared with the 304 matched carriers of pathogenic variants without cancer (OR, 0.62 for ≥6 years of use).[123] Finally, a meta-analysis of 18 studies that included 13,627 carriers of BRCA pathogenic variants, 2,855 of whom had breast cancer and 1,503 of whom had ovarian cancer, reported a significantly reduced risk of ovarian cancer (summary RR, 0.50; 95% CI, 0.33–0.75) associated with OC use. The authors also reported significantly higher risk reductions with longer duration of OC use (36% reduction in risk for each additional 10 years of OC use). There was no association with breast cancer risk and use of OC pills formulated after 1975.[128]

Level of evidence: 3aii

##### Risk-reducing bilateral salpingectomy

Risk-reducing bilateral salpingectomy with delayed oophorectomy has been suggested as an interim procedure to reduce risk in BRCA1/BRCA2 carriers.[129,130] There are no data available on the efficacy of salpingectomy as a risk-reducing procedure. The procedure preserves ovarian function and spares the premenopausal patient the adverse effects of a premature menopause. The procedure can be performed using a minimally invasive approach, and a subsequent bilateral oophorectomy could be deferred until the patient approaches menopause. While the data make a compelling argument that some pelvic serous cancers in carriers of BRCA pathogenic variants originate in the fallopian tube, some cancers clearly arise in the ovary. Furthermore, bilateral salpingectomy could give patients a false sense of security that they have eliminated their cancer risk as completely as if they had undergone a bilateral salpingo-oophorectomy. A small study of 14 young carriers of BRCA pathogenic variants documented the procedure as feasible.[131] However, efficacy and impact on ovarian function was not assessed in this study. Future prospective trials are needed to establish the validity of the procedure as a risk-reducing intervention.

In a statistical Markov model using Monte Carlo simulation, risk-reducing salpingectomy with delayed oophorectomy was a cost-effective strategy considering quality-adjusted life expectancy for women with pathogenic variants in BRCA1/BRCA2.[132] Another study modeling ovarian cancer risk and effects of RRSO and salpingectomy found that the difference in estimated ovarian cancer risk is small when salpingectomy is performed on women of childbearing age and oophorectomy is performed 5 to 10 years later.[133]

Prospective studies are under way evaluating the impact of bilateral salpingectomy with delayed oophorectomy on patient satisfaction and the reduction in ovarian cancer.[134] A prospective, nonrandomized, controlled trial from the Netherlands compared quality of life (QOL) in women who underwent salpingectomy versus those who underwent standard RRSO. After 1 year of follow-up, women whose ovaries were retained had better QOL, even when compared with women who took estrogen after RRSO.[135]

Level of evidence: 4b

#### Screening and surveillance

Effective ovarian cancer screening is particularly important for women carrying pathogenic variants in BRCA1, BRCA2, and mismatch repair genes (e.g., MLH1, MSH2, MSH6, PMS2) because these pathogenic variants increase ovarian cancer risk.

While this is an active area of research with a number of promising new biomarkers in early development, at present, none of these biomarkers alone or in combination have been sufficiently well studied to justify their routine clinical use for screening purposes, either in the general population or in women at increased genetic risk.

Refer to the PDQ summary on Ovarian, Fallopian Tube, and Primary Peritoneal Cancers Screening for information on screening in the general population.

##### Clinical examination

In the general population, clinical examination of the ovaries has neither the specificity nor the sensitivity to reliably identify early-stage ovarian cancer. No data exist regarding the benefit of clinical examination of the ovaries (bimanual pelvic examination) in women at inherited risk of ovarian cancer.

Level of evidence: Insufficient evidence

##### Transvaginal ultrasound (TVUS)

The first prospective study of TVUS and cancer antigen–125 (CA-125) with survival as the primary outcome was completed in 2009. Of the 3,532 high-risk women screened, 981 were carriers of BRCA pathogenic variants, 49 of whom developed ovarian cancer. The 5- and 10-year survival rates were 58.6% (95% CI, 50.9%–66.3%) and 36% (95% CI, 27%–45%), respectively, and there were no differences in survival rates between carriers and noncarriers. A major limitation of the study was the absence of a control group. Despite limitations, this study suggests that annual surveillance by TVUS and CA-125 level appears to be ineffective in detecting tumors at an early stage to substantially influence survival.[136]

In the United Kingdom Familial Ovarian Cancer Screening Study, 3,563 women with an estimated 10% or higher lifetime risk of ovarian cancer were screened with annual ultrasound and serum CA-125 measurements for a mean of 3.2 years. Four of 13 screen-detected cancers were stage I or II. Women screened within the previous year were less likely to have higher than stage IIIC disease; there was also a trend towards better rates of optimal cytoreduction and improved OS. Furthermore, most of the cancers occurred in women with known ovarian cancer susceptibility genes, identifying a cohort at highest cancer risk for consideration of screening.[137] Phase II of this study increased the frequency of screening to every 4 months; the impact of this is not yet available.

Level of evidence: 4

##### Serum CA-125

A novel modification of CA-125 screening is based on the hypothesis that rising CA-125 levels over time may provide better ovarian cancer screening performance characteristics than simply classifying CA-125 as normal or abnormal based on an arbitrary cut-off value. This has been implemented in the form of the risk of ovarian cancer algorithm (ROCA), an investigational statistical model that incorporates serial CA-125 test results and other covariates into a computation that produces an estimate of the likelihood that ovarian cancer is present in the screened subject. The first report of this strategy, based on reanalysis of 5,550 average-risk women from the Stockholm Ovarian Cancer screening trial, suggested that ovarian cancer cases and controls could be distinguished with 99.7% sensitivity, 83% specificity, and a PPV of 16%. That PPV represents an eightfold increase over the 2% PPV reported with a single measure of CA-125.[138] This report was followed by applying the ROCA to 33,621 serial CA-125 values obtained from the 9,233 average-risk postmenopausal women in a prospective British ovarian cancer screening trial.[139] The area under the receiver operator curve increased from 84% to 93% (P = .01) for ROCA compared with a fixed CA-125 cutoff. These observations represented the first evidence that preclinical detection of ovarian cancer might be improved using this screening strategy. A prospective study of 13,000 healthy volunteers aged 50 years and older in England used serial CA-125 values and the ROCA to stratify participants into low, intermediate, and elevated risk subgroups.[140] Each had its own prescribed management strategy, including TVUS and repeat CA-125 either annually (low risk) or at 3 months (intermediate risk). Using this protocol, ROCA was found to have a specificity of 99.8% and a PPV of 19%.

Two prospective trials in England used the ROCA. The United Kingdom Collaborative Trial of Ovarian Cancer Screening (UKCTOCS (https://www.cancer.gov/clinicaltrials/NCT00058032)) randomly assigned normal-risk women to either (1) no screening, (2) annual ultrasound, or (3) multimodal screening (N = 202,638; accrual completed; follow-up ended in 2014), and the U.K. Familial Ovarian Cancer Screening Study (UKFOCSS (https://www.cancer.gov/clinicaltrials/NCT00033488)) targeted high-risk women (accrual completed). There are also two high-risk cohorts using the ROCA under evaluation in the United States: the Cancer Genetics Network ROCA Study (N = 2,500; follow-up complete; analysis under way) and the Gynecologic Oncology Group Protocol 199 (GOG-0199 (https://www.cancer.gov/clinicaltrials/NCT00043472); enrollment complete; follow-up ended in 2011).[141] Thus, additional data regarding the utility of this currently investigational screening strategy will become available.

Level of evidence: 4

### HRT in Carriers of BRCA1/2 Pathogenic Variants

The effect of HRT on breast cancer risk among carriers of a BRCA1 or BRCA2 pathogenic variant has been examined in two studies. In a prospective study of 462 carriers of BRCA1 and BRCA2 pathogenic variants, bilateral RRSO (n = 155) was significantly associated with breast cancer risk-reduction overall (HR, 0.40; 95% CI, 0.18–0.92). When carriers of pathogenic variants without bilateral RRSO or HRT were used as the comparison group, HRT use (n = 93) did not significantly alter the reduction in breast cancer risk associated with bilateral RRSO (HR, 0.37; 95% CI, 0.14–0.96).[142] In a matched case-control study of 472 postmenopausal women with BRCA1 pathogenic variants, HRT use was associated with an overall reduction in breast cancer risk (OR, 0.58; 95% CI, 0.35–0.96; P = .03). A nonsignificant reduction in risk was observed both in women who had undergone bilateral oophorectomy and in those who had not. Women taking estrogen alone had an OR of 0.51 (95% CI, 0.27–0.98; P = .04), while the association with estrogen and progesterone was not statistically significant (OR, 0.66; 95% CI, 0.34–1.27; P = .21).[143] A case-control study of 432 matched pairs of postmenopausal women with a BRCA1 pathogenic variant who had a personal history of cancer were compared with unaffected BRCA1 carriers. The use of HRT was not associated with an increased risk of developing breast cancer (OR, 0.80; P = .24).[144] Especially given the differences in estimated risks associated with HRT between observational studies and the Women's Health Initiative (WHI), these findings should be confirmed in randomized prospective studies,[145] but they suggest that HRT in carriers of BRCA1/BRCA2 pathogenic variants neither increases breast cancer risk nor negates the protective effect of oophorectomy.

Level of evidence: 3aii

### Male Breast Cancer Screening and Surveillance for BRCA1/2 Carriers

Male breast cancer patients have historically presented with advanced-stage disease, which was thought to occur due to a lack of screening. While data on breast cancer screening (via mammogram) in men with inherited risk is limited, recent studies have suggested that the detection rate for male breast cancer is similar to or better than detection rates for breast cancer in women at population risk.[146-148] Specifically, 41 breast cancers were diagnosed in 1,869 men (median age, 55 y; range, 18–96 y) who underwent 2,052 mammograms at a single institution.[146] Participants included 165 men who underwent screening mammograms due to the following: (1) personal or family histories of breast cancer, or (2) genetic predispositions to breast cancer. In these individuals, five node-negative cancers were detected, yielding a cancer detection rate of 18 cancers per 1,000 examinations. In comparison, 36 cancers were diagnosed on 1,781 diagnostic exams performed on symptomatic men with a cancer detection rate of 20 cancers per 1,000 examinations. In 24 of these 36 cases the researchers had records about the cancer diagnoses (i.e., tumor type, tumor size, status of lymph nodes, etc.). These 24 cases had tumors that measured an average of 2.1 cm, and most of the tumors had nodal metastases. Mammography sensitivity, mammography specificity, and PPV of breast biopsies were 100%, 95%, and 50%, respectively. In another cohort, 806 screening mammograms were conducted in 163 asymptomatic males at increased risk for breast cancer based on personal and/or family histories of breast cancer or genetic predispositions.[147] The breast cancer detection rate was reported as 4.9 cancers per 1,000 examinations, which is similar to the cancer detection rate for screening mammography in women (5.4 cancers per 1,000 examinations). Collectively, these studies suggest that screening mammography may help detect breast cancer in males with increased breast cancer risk. Of note, gynecomastia is not a risk factor for male breast cancer, and screening based on the presence of gynecomastia is not recommended.[149]

NCCN guidelines recommend that men with a BRCA pathogenic variant learn how to perform BSEs at age 35 years.[16] CBEs are also recommended every 12 months, beginning at age 35 years. NCCN guidelines recommend that annual mammogram screenings be considered in male BRCA1/2 carriers, especially in BRCA2 carriers. Screening is recommended to begin at age 50 years or 10 years prior to the youngest known male breast cancer in the family (whichever comes first).

### Prostate Cancer Screening and Surveillance for BRCA1/2 Carriers

For more information, see the Screening in carriers of BRCA pathogenic variants section in Genetics of Prostate Cancer.

### Management Guidelines for BRCA1/2 Carriers

Table 3 lists several organizations that have published recommendations for cancer risk assessment and genetic counseling, genetic testing, and/or management for hereditary breast and ovarian cancers.

Table 3. Available Clinical Practice Guidelines for Hereditary Breast and Ovarian Cancer (HBOC)

Organization | Referral Recommendations | Risk Assessment and Genetic Counseling Recommendations | Genetic Testing Recommendations | Management Recommendations
ACMG/NSGC (2015 and 2019) [150,151] | Addressed | Risk Assessment: Addressed | Not addressed | Not addressed
ACMG/NSGC (2015 and 2019) [150,151] | Addressed | Genetic Counseling: Addressed | Not addressed | Not addressed
ACOG (2017) [152] | Addressed | Risk Assessment: Addressed | Addressed | Addressed
ACOG (2017) [152] | Addressed | Genetic Counseling: Addressed | Addressed | Addressed
ASCO (2015) [153] | Not addressed | Risk Assessment: General recommendations; not specific to HBOC | General recommendations; not specific to HBOC | Not addressed
ASCO (2015) [153] | Not addressed | Genetic Counseling: Addressed | General recommendations; not specific to HBOC | Not addressed
ESMO (2023) [154] | Refers to other published guidelines | Risk Assessment: Refers to other published guidelines | Addressed | Addressed
ESMO (2023) [154] | Refers to other published guidelines | Genetic Counseling: Addressed | Addressed | Addressed
NSGC (2021) [155] | Addressed | Risk Assessment: Addressed | Addressed | Refers to other published guidelines
NSGC (2021) [155] | Addressed | Genetic Counseling: Addressed | Addressed | Refers to other published guidelines
NCCN (2024) [16] | Addressed | Risk Assessment: Addressed | Addressed | Addressed
NCCN (2024) [16] | Addressed | Genetic Counseling: Addressed | Addressed | Addressed
SGO (2015, 2017) [152,156] | Addressed | Risk Assessment: Addressed | Addressed | Addressed
SGO (2015, 2017) [152,156] | Addressed | Genetic Counseling: Addressed | Addressed | Addressed
USPSTF^a^ (2019) [157] | Addressed | Risk Assessment: Addressed | Addressed in general terms and other guidelines referenced | Addressed in general terms and other guidelines referenced
USPSTF^a^ (2019) [157] | Addressed | Genetic Counseling: Addressed | Addressed in general terms and other guidelines referenced | Addressed in general terms and other guidelines referenced

ACMG/NSGC = American College of Medical Genetics and Genomics/National Society of Genetic Counselors; ACOG = American College of Obstetricians and Gynecologists; ASCO = American Society of Clinical Oncology; ESMO = European Society for Medical Oncology; NAPBC = National Accreditation Program for Breast Centers; NCCN = National Comprehensive Cancer Network; NSGC = National Society of Genetic Counselors; SGO = Society of Gynecologic Oncology; USPSTF = U.S. Preventive Services Task Force.

^a^The USPSTF guidelines apply to individuals without a prior cancer diagnosis.

### References

U.S. Preventive Services Task Force: Genetic risk assessment and BRCA mutation testing for breast and ovarian cancer susceptibility: recommendation statement. Ann Intern Med 143 (5): 355-61, 2005.16144894
Domchek SM, Friebel TM, Singer CF, et al.: Association of risk-reducing surgery in BRCA1 or BRCA2 mutation carriers with cancer risk and mortality. JAMA 304 (9): 967-75, 2010.20810374
Rebbeck TR, Friebel T, Lynch HT, et al.: Bilateral prophylactic mastectomy reduces breast cancer risk in BRCA1 and BRCA2 mutation carriers: the PROSE Study Group. J Clin Oncol 22 (6): 1055-62, 2004.14981104
Evans DG, Ingham SL, Baildam A, et al.: Contralateral mastectomy improves survival in women with BRCA1/2-associated breast cancer. Breast Cancer Res Treat 140 (1): 135-42, 2013.23784379
Kurian AW, Sigal BM, Plevritis SK: Survival analysis of cancer risk reduction strategies for BRCA1/2 mutation carriers. J Clin Oncol 28 (2): 222-31, 2010.19996031
Kauff ND, Domchek SM, Friebel TM, et al.: Risk-reducing salpingo-oophorectomy for the prevention of BRCA1- and BRCA2-associated breast and gynecologic cancer: a multicenter, prospective study. J Clin Oncol 26 (8): 1331-7, 2008.18268356
Finch AP, Lubinski J, Møller P, et al.: Impact of oophorectomy on cancer incidence and mortality in women with a BRCA1 or BRCA2 mutation. J Clin Oncol 32 (15): 1547-53, 2014.24567435
Sardanelli F, Podo F, D'Agnolo G, et al.: Multicenter comparative multimodality surveillance of women at genetic-familial high risk for breast cancer (HIBCRIT study): interim results. Radiology 242 (3): 698-715, 2007.17244718
Narod SA, Lubinski J, Ghadirian P, et al.: Screening mammography and risk of breast cancer in BRCA1 and BRCA2 mutation carriers: a case-control study. Lancet Oncol 7 (5): 402-6, 2006.16648044
Goldfrank D, Chuai S, Bernstein JL, et al.: Effect of mammography on breast cancer risk in women with mutations in BRCA1 or BRCA2. Cancer Epidemiol Biomarkers Prev 15 (11): 2311-3, 2006.17119064
Giannakeas V, Lubinski J, Gronwald J, et al.: Mammography screening and the risk of breast cancer in BRCA1 and BRCA2 mutation carriers: a prospective study. Breast Cancer Res Treat 147 (1): 113-8, 2014.25082516
Andrieu N, Easton DF, Chang-Claude J, et al.: Effect of chest X-rays on the risk of breast cancer among BRCA1/2 mutation carriers in the international BRCA1/2 carrier cohort study: a report from the EMBRACE, GENEPSO, GEO-HEBON, and IBCCS Collaborators' Group. J Clin Oncol 24 (21): 3361-6, 2006.16801631
Pijpe A, Andrieu N, Easton DF, et al.: Exposure to diagnostic radiation and risk of breast cancer among carriers of BRCA1/2 mutations: retrospective cohort study (GENE-RAD-RISK). BMJ 345: e5660, 2012.22956590
Berrington de Gonzalez A, Berg CD, Visvanathan K, et al.: Estimated risk of radiation-induced breast cancer from mammographic screening for young BRCA mutation carriers. J Natl Cancer Inst 101 (3): 205-9, 2009.19176458
Lowry KP, Lee JM, Kong CY, et al.: Annual screening strategies in BRCA1 and BRCA2 gene mutation carriers: a comparative effectiveness analysis. Cancer 118 (8): 2021-30, 2012.21935911
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Breast, Ovarian, and Pancreatic. Version 2.2024. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2023. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_bop.pdf) Last accessed September 18, 2024.
Kriege M, Brekelmans CT, Boetes C, et al.: Efficacy of MRI and mammography for breast-cancer screening in women with a familial or genetic predisposition. N Engl J Med 351 (5): 427-37, 2004.15282350
Kuhl C, Weigel S, Schrading S, et al.: Prospective multicenter cohort study to refine management recommendations for women at elevated familial risk of breast cancer: the EVA trial. J Clin Oncol 28 (9): 1450-7, 2010.20177029
Rijnsburger AJ, Obdeijn IM, Kaas R, et al.: BRCA1-associated breast cancers present differently from BRCA2-associated and familial cases: long-term follow-up of the Dutch MRISC Screening Study. J Clin Oncol 28 (36): 5265-73, 2010.21079137
Warner E, Plewes DB, Hill KA, et al.: Surveillance of BRCA1 and BRCA2 mutation carriers with magnetic resonance imaging, ultrasound, mammography, and clinical breast examination. JAMA 292 (11): 1317-25, 2004.15367553
Leach MO, Boggis CR, Dixon AK, et al.: Screening with magnetic resonance imaging and mammography of a UK population at high familial risk of breast cancer: a prospective multicentre cohort study (MARIBS). Lancet 365 (9473): 1769-78, 2005 May 21-27.15910949
Weinstein SP, Localio AR, Conant EF, et al.: Multimodality screening of high-risk women: a prospective cohort study. J Clin Oncol 27 (36): 6124-8, 2009.19884532
Sardanelli F, Podo F, Santoro F, et al.: Multicenter surveillance of women at high genetic breast cancer risk using mammography, ultrasonography, and contrast-enhanced magnetic resonance imaging (the high breast cancer risk italian 1 study): final results. Invest Radiol 46 (2): 94-105, 2011.21139507
Lord SJ, Lei W, Craft P, et al.: A systematic review of the effectiveness of magnetic resonance imaging (MRI) as an addition to mammography and ultrasound in screening young women at high risk of breast cancer. Eur J Cancer 43 (13): 1905-17, 2007.17681781
Obdeijn IM, Loo CE, Rijnsburger AJ, et al.: Assessment of false-negative cases of breast MR imaging in women with a familial or genetic predisposition. Breast Cancer Res Treat 119 (2): 399-407, 2010.19876732
Saslow D, Boetes C, Burke W, et al.: American Cancer Society guidelines for breast screening with MRI as an adjunct to mammography. CA Cancer J Clin 57 (2): 75-89, 2007 Mar-Apr.17392385
Shah P, Rosen M, Stopfer J, et al.: Prospective study of breast MRI in BRCA1 and BRCA2 mutation carriers: effect of mutation status on cancer incidence. Breast Cancer Res Treat 118 (3): 539-46, 2009.19609668
Golan O, Amitai Y, Barnea Y, et al.: Yield of surveillance magnetic resonance imaging after bilateral mastectomy and reconstruction: a retrospective cohort study. Breast Cancer Res Treat 174 (2): 463-468, 2019.30511241
O'Driscoll D, Warren R, MacKay J, et al.: Screening with breast ultrasound in a population at moderate risk due to family history. J Med Screen 8 (2): 106-9, 2001.11480440 21372763
Lehman CD, Isaacs C, Schnall MD, et al.: Cancer yield of mammography, MR, and US in high-risk women: prospective multi-institution breast cancer screening study. Radiology 244 (2): 381-8, 2007.17641362
McGee J, Giannakeas V, Karlan B, et al.: Risk of breast cancer after a diagnosis of ovarian cancer in BRCA mutation carriers: Is preventive mastectomy warranted? Gynecol Oncol 145 (2): 346-351, 2017.28314588
Hartmann LC, Sellers TA, Schaid DJ, et al.: Efficacy of bilateral prophylactic mastectomy in BRCA1 and BRCA2 gene mutation carriers. J Natl Cancer Inst 93 (21): 1633-7, 2001.11698567 21555269
Meijers-Heijboer H, van Geel B, van Putten WL, et al.: Breast cancer after prophylactic bilateral mastectomy in women with a BRCA1 or BRCA2 mutation. N Engl J Med 345 (3): 159-64, 2001.11463009 21333044
Hartmann LC, Schaid DJ, Woods JE, et al.: Efficacy of bilateral prophylactic mastectomy in women with a family history of breast cancer. N Engl J Med 340 (2): 77-84, 1999.9887158 99091091
Kurian AW, Munoz DF, Rust P, et al.: Online tool to guide decisions for BRCA1/2 mutation carriers. J Clin Oncol 30 (5): 497-506, 2012.22231042
Nichols HB, Berrington de González A, Lacey JV, et al.: Declining incidence of contralateral breast cancer in the United States from 1975 to 2006. J Clin Oncol 29 (12): 1564-9, 2011.21402610
Fayanju OM, Stoll CR, Fowler S, et al.: Contralateral prophylactic mastectomy after unilateral breast cancer: a systematic review and meta-analysis. Ann Surg 260 (6): 1000-10, 2014.24950272
Metcalfe K, Gershman S, Ghadirian P, et al.: Contralateral mastectomy and survival after breast cancer in carriers of BRCA1 and BRCA2 mutations: retrospective analysis. BMJ 348: g226, 2014.24519767
Chiba A, Hoskin TL, Hallberg EJ, et al.: Impact that Timing of Genetic Mutation Diagnosis has on Surgical Decision Making and Outcome for BRCA1/BRCA2 Mutation Carriers with Breast Cancer. Ann Surg Oncol 23 (10): 3232-8, 2016.27338744
Heemskerk-Gerritsen BA, Rookus MA, Aalfs CM, et al.: Improved overall survival after contralateral risk-reducing mastectomy in BRCA1/2 mutation carriers with a history of unilateral breast cancer: a prospective analysis. Int J Cancer 136 (3): 668-77, 2015.24947112
Jatoi I, Parsons HM: Contralateral prophylactic mastectomy and its association with reduced mortality: evidence for selection bias. Breast Cancer Res Treat 148 (2): 389-96, 2014.25301088
Yao K, Liederbach E, Tang R, et al.: Nipple-sparing mastectomy in BRCA1/2 mutation carriers: an interim analysis and review of the literature. Ann Surg Oncol 22 (2): 370-6, 2015.25023546
Manning AT, Wood C, Eaton A, et al.: Nipple-sparing mastectomy in patients with BRCA1/2 mutations and variants of uncertain significance. Br J Surg 102 (11): 1354-9, 2015.26313374
Jakub JW, Peled AW, Gray RJ, et al.: Oncologic Safety of Prophylactic Nipple-Sparing Mastectomy in a Population With BRCA Mutations: A Multi-institutional Study. JAMA Surg 153 (2): 123-129, 2018.28903167
Kauff ND, Brogi E, Scheuer L, et al.: Epithelial lesions in prophylactic mastectomy specimens from women with BRCA mutations. Cancer 97 (7): 1601-8, 2003.12655515
Hoogerbrugge N, Bult P, de Widt-Levert LM, et al.: High prevalence of premalignant lesions in prophylactically removed breasts from women at hereditary risk for breast cancer. J Clin Oncol 21 (1): 41-5, 2003.12506168 22393555
Kroiss R, Winkler V, Kalteis K, et al.: Prevalence of pre-malignant and malignant lesions in prophylactic mastectomy specimens of BRCA1 mutation carriers: comparison with a control group. J Cancer Res Clin Oncol 134 (10): 1113-21, 2008.18392852
Scott CI, Iorgulescu DG, Thorne HJ, et al.: Clinical, pathological and genetic features of women at high familial risk of breast cancer undergoing prophylactic mastectomy. Clin Genet 64 (2): 111-21, 2003.12859406
Olson JE, Sellers TA, Iturria SJ, et al.: Bilateral oophorectomy and breast cancer risk reduction among women with a family history. Cancer Detect Prev 28 (5): 357-60, 2004.15542261
Rebbeck TR, Kauff ND, Domchek SM: Meta-analysis of risk reduction estimates associated with risk-reducing salpingo-oophorectomy in BRCA1 or BRCA2 mutation carriers. J Natl Cancer Inst 101 (2): 80-7, 2009.19141781
Heemskerk-Gerritsen BA, Seynaeve C, van Asperen CJ, et al.: Breast cancer risk after salpingo-oophorectomy in healthy BRCA1/2 mutation carriers: revisiting the evidence for risk reduction. J Natl Cancer Inst 107 (5): , 2015.25788320
Chai X, Domchek S, Kauff N, et al.: RE: Breast Cancer Risk After Salpingo-Oophorectomy in Healthy BRCA1/2 Mutation Carriers: Revisiting the Evidence for Risk Reduction. J Natl Cancer Inst 107 (9): , 2015.26264690
Metcalfe K, Lynch HT, Foulkes WD, et al.: Effect of Oophorectomy on Survival After Breast Cancer in BRCA1 and BRCA2 Mutation Carriers. JAMA Oncol 1 (3): 306-13, 2015.26181175
Kotsopoulos J, Huzarski T, Gronwald J, et al.: Bilateral Oophorectomy and Breast Cancer Risk in BRCA1 and BRCA2 Mutation Carriers. J Natl Cancer Inst 109 (1): , 2017.27601060
Terry MB, Daly MB, Phillips KA, et al.: Risk-Reducing Oophorectomy and Breast Cancer Risk Across the Spectrum of Familial Risk. J Natl Cancer Inst 111 (3): 331-334, 2019.30496449
Marchetti C, De Felice F, Palaia I, et al.: Risk-reducing salpingo-oophorectomy: a meta-analysis on impact on ovarian cancer risk and all cause mortality in BRCA 1 and BRCA 2 mutation carriers. BMC Womens Health 14: 150, 2014.25494812
Fisher B, Costantino JP, Wickerham DL, et al.: Tamoxifen for prevention of breast cancer: report of the National Surgical Adjuvant Breast and Bowel Project P-1 Study. J Natl Cancer Inst 90 (18): 1371-88, 1998.9747868 98418640
Veronesi U, Maisonneuve P, Costa A, et al.: Prevention of breast cancer with tamoxifen: preliminary findings from the Italian randomised trial among hysterectomised women. Italian Tamoxifen Prevention Study. Lancet 352 (9122): 93-7, 1998.9672273 98336017
Powles T, Eeles R, Ashley S, et al.: Interim analysis of the incidence of breast cancer in the Royal Marsden Hospital tamoxifen randomised chemoprevention trial. Lancet 352 (9122): 98-101, 1998.9672274 98336018
Cuzick J, Sestak I, Cawthorn S, et al.: Tamoxifen for prevention of breast cancer: extended long-term follow-up of the IBIS-I breast cancer prevention trial. Lancet Oncol 16 (1): 67-75, 2015.25497694
King MC, Wieand S, Hale K, et al.: Tamoxifen and breast cancer incidence among women with inherited mutations in BRCA1 and BRCA2: National Surgical Adjuvant Breast and Bowel Project (NSABP-P1) Breast Cancer Prevention Trial. JAMA 286 (18): 2251-6, 2001.11710890 21568414
Narod SA, Brunet JS, Ghadirian P, et al.: Tamoxifen and risk of contralateral breast cancer in BRCA1 and BRCA2 mutation carriers: a case-control study. Hereditary Breast Cancer Clinical Study Group. Lancet 356 (9245): 1876-81, 2000.11130383
Pierce LJ, Levin AM, Rebbeck TR, et al.: Ten-year multi-institutional results of breast-conserving surgery and radiotherapy in BRCA1/2-associated stage I/II breast cancer. J Clin Oncol 24 (16): 2437-43, 2006.16636335
Gronwald J, Tung N, Foulkes WD, et al.: Tamoxifen and contralateral breast cancer in BRCA1 and BRCA2 carriers: an update. Int J Cancer 118 (9): 2281-4, 2006.16331614
Phillips KA, Milne RL, Rookus MA, et al.: Tamoxifen and risk of contralateral breast cancer for BRCA1 and BRCA2 mutation carriers. J Clin Oncol 31 (25): 3091-9, 2013.23918944
Vogel VG, Costantino JP, Wickerham DL, et al.: Effects of tamoxifen vs raloxifene on the risk of developing invasive breast cancer and other disease outcomes: the NSABP Study of Tamoxifen and Raloxifene (STAR) P-2 trial. JAMA 295 (23): 2727-41, 2006.16754727
Land SR, Wickerham DL, Costantino JP, et al.: Patient-reported symptoms and quality of life during treatment with tamoxifen or raloxifene for breast cancer prevention: the NSABP Study of Tamoxifen and Raloxifene (STAR) P-2 trial. JAMA 295 (23): 2742-51, 2006.16754728
Reding KW, Bernstein JL, Langholz BM, et al.: Adjuvant systemic therapy for breast cancer in BRCA1/BRCA2 mutation carriers in a population-based study of risk of contralateral breast cancer. Breast Cancer Res Treat 123 (2): 491-8, 2010.20135344
Vicus D, Rosen B, Lubinski J, et al.: Tamoxifen and the risk of ovarian cancer in BRCA1 mutation carriers. Gynecol Oncol 115 (1): 135-7, 2009.19577280
Kauff ND, Satagopan JM, Robson ME, et al.: Risk-reducing salpingo-oophorectomy in women with a BRCA1 or BRCA2 mutation. N Engl J Med 346 (21): 1609-15, 2002.12023992 22022073
Kotsopoulos J, Lubinski J, Lynch HT, et al.: Oophorectomy after menopause and the risk of breast cancer in BRCA1 and BRCA2 mutation carriers. Cancer Epidemiol Biomarkers Prev 21 (7): 1089-96, 2012.22564871
Domchek SM, Friebel TM, Neuhausen SL, et al.: Mortality after bilateral salpingo-oophorectomy in BRCA1 and BRCA2 mutation carriers: a prospective cohort study. Lancet Oncol 7 (3): 223-9, 2006.16510331
Leeper K, Garcia R, Swisher E, et al.: Pathologic findings in prophylactic oophorectomy specimens in high-risk women. Gynecol Oncol 87 (1): 52-6, 2002.12468342
Olivier RI, van Beurden M, Lubsen MA, et al.: Clinical outcome of prophylactic oophorectomy in BRCA1/BRCA2 mutation carriers and events during follow-up. Br J Cancer 90 (8): 1492-7, 2004.15083174
Colgan TJ, Murphy J, Cole DE, et al.: Occult carcinoma in prophylactic oophorectomy specimens: prevalence and association with BRCA germline mutation status. Am J Surg Pathol 25 (10): 1283-9, 2001.11688463
Powell CB, Kenley E, Chen LM, et al.: Risk-reducing salpingo-oophorectomy in BRCA mutation carriers: role of serial sectioning in the detection of occult malignancy. J Clin Oncol 23 (1): 127-32, 2005.15625367
Callahan MJ, Crum CP, Medeiros F, et al.: Primary fallopian tube malignancies in BRCA-positive women undergoing surgery for ovarian cancer risk reduction. J Clin Oncol 25 (25): 3985-90, 2007.17761984
Domchek SM, Friebel TM, Garber JE, et al.: Occult ovarian cancers identified at risk-reducing salpingo-oophorectomy in a prospective cohort of BRCA1/2 mutation carriers. Breast Cancer Res Treat 124 (1): 195-203, 2010.20180014
Powell CB, Chen LM, McLennan J, et al.: Risk-reducing salpingo-oophorectomy (RRSO) in BRCA mutation carriers: experience with a consecutive series of 111 patients using a standardized surgical-pathological protocol. Int J Gynecol Cancer 21 (5): 846-51, 2011.21670699
Scheuer L, Kauff N, Robson M, et al.: Outcome of preventive surgery and screening for breast and ovarian cancer in BRCA mutation carriers. J Clin Oncol 20 (5): 1260-8, 2002.11870168 21859408
Rush SK, Swisher EM, Garcia RL, et al.: Pathologic findings and clinical outcomes in women undergoing risk-reducing surgery to prevent ovarian and fallopian tube carcinoma: A large prospective single institution experience. Gynecol Oncol 157 (2): 514-520, 2020.32199636
Piedimonte S, Frank C, Laprise C, et al.: Occult Tubal Carcinoma After Risk-Reducing Salpingo-oophorectomy: A Systematic Review. Obstet Gynecol 135 (3): 498-508, 2020.32028491
Sherman ME, Piedmonte M, Mai PL, et al.: Pathologic findings at risk-reducing salpingo-oophorectomy: primary results from Gynecologic Oncology Group Trial GOG-0199. J Clin Oncol 32 (29): 3275-83, 2014.25199754
Crosbie EJ, Flaum N, Harkness EF, et al.: Specialist oncological surgery for removal of the ovaries and fallopian tubes in BRCA1 and BRCA2 pathogenic variant carriers may reduce primary peritoneal cancer risk to very low levels. Int J Cancer 148 (5): 1155-1163, 2021.33152107
Paley PJ, Swisher EM, Garcia RL, et al.: Occult cancer of the fallopian tube in BRCA-1 germline mutation carriers at prophylactic oophorectomy: a case for recommending hysterectomy at surgical prophylaxis. Gynecol Oncol 80 (2): 176-80, 2001.11161856 21100557
Rose PG, Shrigley R, Wiesner GL: Germline BRCA2 mutation in a patient with fallopian tube carcinoma: a case report. Gynecol Oncol 77 (2): 319-20, 2000.10785486
Zweemer RP, van Diest PJ, Verheijen RH, et al.: Molecular evidence linking primary cancer of the fallopian tube to BRCA1 germline mutations. Gynecol Oncol 76 (1): 45-50, 2000.10620440
Piek JM, Torrenga B, Hermsen B, et al.: Histopathological characteristics of BRCA1- and BRCA2-associated intraperitoneal cancer: a clinic-based study. Fam Cancer 2 (2): 73-8, 2003.14574155
Levine DA, Argenta PA, Yee CJ, et al.: Fallopian tube and primary peritoneal carcinomas associated with BRCA mutations. J Clin Oncol 21 (22): 4222-7, 2003.14615451
Aziz S, Kuperstein G, Rosen B, et al.: A genetic epidemiological study of carcinoma of the fallopian tube. Gynecol Oncol 80 (3): 341-5, 2001.11263928
Piek JM, van Diest PJ, Zweemer RP, et al.: Dysplastic changes in prophylactically removed Fallopian tubes of women predisposed to developing ovarian cancer. J Pathol 195 (4): 451-6, 2001.11745677
Kindelberger DW, Lee Y, Miron A, et al.: Intraepithelial carcinoma of the fimbria and pelvic serous carcinoma: Evidence for a causal relationship. Am J Surg Pathol 31 (2): 161-9, 2007.17255760
Rabban JT, Krasik E, Chen LM, et al.: Multistep level sections to detect occult fallopian tube carcinoma in risk-reducing salpingo-oophorectomies from women with BRCA mutations: implications for defining an optimal specimen dissection protocol. Am J Surg Pathol 33 (12): 1878-85, 2009.19898224
Society of Gynecologic Oncologists Clinical Practice Committee Statement on Prophylactic Salpingo-oophorectomy. Gynecol Oncol 98 (2): 179-81, 2005.15979696
Steenbeek MP, van Bommel MHD, Bulten J, et al.: Risk of Peritoneal Carcinomatosis After Risk-Reducing Salpingo-Oophorectomy: A Systematic Review and Individual Patient Data Meta-Analysis. J Clin Oncol 40 (17): 1879-1891, 2022.35302882
Piver MS, Jishi MF, Tsukada Y, et al.: Primary peritoneal carcinoma after prophylactic oophorectomy in women with a family history of ovarian cancer. A report of the Gilda Radner Familial Ovarian Cancer Registry. Cancer 71 (9): 2751-5, 1993.8467455 93223130
Casey MJ, Synder C, Bewtra C, et al.: Intra-abdominal carcinomatosis after prophylactic oophorectomy in women of hereditary breast ovarian cancer syndrome kindreds associated with BRCA1 and BRCA2 mutations. Gynecol Oncol 97 (2): 457-67, 2005.15863145
Finch A, Beiner M, Lubinski J, et al.: Salpingo-oophorectomy and the risk of ovarian, fallopian tube, and peritoneal cancers in women with a BRCA1 or BRCA2 Mutation. JAMA 296 (2): 185-92, 2006.16835424
Powell CB, Swisher EM, Cass I, et al.: Long term follow up of BRCA1 and BRCA2 mutation carriers with unsuspected neoplasia identified at risk reducing salpingo-oophorectomy. Gynecol Oncol 129 (2): 364-71, 2013.23391663
Cowan R, Nobre SP, Pradhan N, et al.: Outcomes of incidentally detected ovarian cancers diagnosed at time of risk-reducing salpingo-oophorectomy in BRCA mutation carriers. Gynecol Oncol 161 (2): 521-526, 2021.33712278
Zakhour M, Danovitch Y, Lester J, et al.: Occult and subsequent cancer incidence following risk-reducing surgery in BRCA mutation carriers. Gynecol Oncol 143 (2): 231-235, 2016.27623252
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Breast, Ovarian, and Pancreatic. Version 1.2023. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2022. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_bop.pdf) Last accessed June 24, 2024.
Chen S, Iversen ES, Friebel T, et al.: Characterization of BRCA1 and BRCA2 mutations in a large United States sample. J Clin Oncol 24 (6): 863-71, 2006.16484695
Antoniou A, Pharoah PD, Narod S, et al.: Average risks of breast and ovarian cancer associated with BRCA1 or BRCA2 mutations detected in case Series unselected for family history: a combined analysis of 22 studies. Am J Hum Genet 72 (5): 1117-30, 2003.12677558 22589965
Solsky I, Chen J, Rebbeck TR: Precision prophylaxis: Identifying the optimal timing for risk-reducing salpingo-oophorectomy based on type of BRCA1 and BRCA2 cluster region mutations. Gynecol Oncol 156 (2): 363-376, 2020.31918993
Lavie O, Hornreich G, Ben-Arie A, et al.: BRCA germline mutations in Jewish women with uterine serous papillary carcinoma. Gynecol Oncol 92 (2): 521-4, 2004.14766242
Goshen R, Chu W, Elit L, et al.: Is uterine papillary serous adenocarcinoma a manifestation of the hereditary breast-ovarian cancer syndrome? Gynecol Oncol 79 (3): 477-81, 2000.11104623
Beiner ME, Finch A, Rosen B, et al.: The risk of endometrial cancer in women with BRCA1 and BRCA2 mutations. A prospective study. Gynecol Oncol 104 (1): 7-10, 2007.16962648
Segev Y, Iqbal J, Lubinski J, et al.: The incidence of endometrial cancer in women with BRCA1 and BRCA2 mutations: an international prospective cohort study. Gynecol Oncol 130 (1): 127-31, 2013.23562522
Levine DA, Lin O, Barakat RR, et al.: Risk of endometrial carcinoma associated with BRCA mutation. Gynecol Oncol 80 (3): 395-8, 2001.11263938
Lu KH, Kauff ND: Does a BRCA mutation plus tamoxifen equal hysterectomy? Gynecol Oncol 104 (1): 3-4, 2007.17222708
Mejia-Gomez J, Gronwald J, Senter L, et al.: Factors associated with use of hormone therapy after preventive oophorectomy in BRCA mutation carriers. Menopause 27 (12): 1396-1402, 2020.32796289
Madalinska JB, Hollenstein J, Bleiker E, et al.: Quality-of-life effects of prophylactic salpingo-oophorectomy versus gynecologic screening among women at increased risk of hereditary ovarian cancer. J Clin Oncol 23 (28): 6890-8, 2005.16129845
Rocca WA, Grossardt BR, de Andrade M, et al.: Survival patterns after oophorectomy in premenopausal women: a population-based cohort study. Lancet Oncol 7 (10): 821-8, 2006.17012044
Rocca WA, Bower JH, Maraganore DM, et al.: Increased risk of parkinsonism in women who underwent oophorectomy before menopause. Neurology 70 (3): 200-9, 2008.17761549
Shuster LT, Rhodes DJ, Gostout BS, et al.: Premature menopause or early menopause: long-term health consequences. Maturitas 65 (2): 161-6, 2010.19733988
Parker WH, Broder MS, Chang E, et al.: Ovarian conservation at the time of hysterectomy and long-term health outcomes in the nurses' health study. Obstet Gynecol 113 (5): 1027-37, 2009.19384117
Rivera CM, Grossardt BR, Rhodes DJ, et al.: Increased cardiovascular mortality after early bilateral oophorectomy. Menopause 16 (1): 15-23, 2009 Jan-Feb.19034050
Michelsen TM, Pripp AH, Tonstad S, et al.: Metabolic syndrome after risk-reducing salpingo-oophorectomy in women at high risk for hereditary breast ovarian cancer: a controlled observational study. Eur J Cancer 45 (1): 82-9, 2009.19008092
Collaborative Group on Epidemiological Studies of Ovarian Cancer, Beral V, Doll R, et al.: Ovarian cancer and oral contraceptives: collaborative reanalysis of data from 45 epidemiological studies including 23,257 women with ovarian cancer and 87,303 controls. Lancet 371 (9609): 303-14, 2008.18294997
Narod SA, Risch H, Moslehi R, et al.: Oral contraceptives and the risk of hereditary ovarian cancer. Hereditary Ovarian Cancer Clinical Study Group. N Engl J Med 339 (7): 424-8, 1998.9700175 98355342
Narod SA, Sun P, Ghadirian P, et al.: Tubal ligation and risk of ovarian cancer in carriers of BRCA1 or BRCA2 mutations: a case-control study. Lancet 357 (9267): 1467-70, 2001.11377596 21272935
Whittemore AS, Balise RR, Pharoah PD, et al.: Oral contraceptive use and ovarian cancer risk among carriers of BRCA1 or BRCA2 mutations. Br J Cancer 91 (11): 1911-5, 2004.15545966
McGuire V, Felberg A, Mills M, et al.: Relation of contraceptive and reproductive history to ovarian cancer risk in carriers and noncarriers of BRCA1 gene mutations. Am J Epidemiol 160 (7): 613-8, 2004.15383404
McLaughlin JR, Risch HA, Lubinski J, et al.: Reproductive risk factors for ovarian cancer in carriers of BRCA1 or BRCA2 mutations: a case-control study. Lancet Oncol 8 (1): 26-34, 2007.17196508
Modan B, Hartge P, Hirsh-Yechezkel G, et al.: Parity, oral contraceptives, and the risk of ovarian cancer among carriers and noncarriers of a BRCA1 or BRCA2 mutation. N Engl J Med 345 (4): 235-40, 2001.11474660 21342634
Kotsopoulos J, Lubinski J, Gronwald J, et al.: Factors influencing ovulation and the risk of ovarian cancer in BRCA1 and BRCA2 mutation carriers. Int J Cancer 137 (5): 1136-46, 2015.25482078
Iodice S, Barile M, Rotmensz N, et al.: Oral contraceptive use and breast or ovarian cancer risk in BRCA1/2 carriers: a meta-analysis. Eur J Cancer 46 (12): 2275-84, 2010.20537530
Greene MH, Mai PL, Schwartz PE: Does bilateral salpingectomy with ovarian retention warrant consideration as a temporary bridge to risk-reducing bilateral oophorectomy in BRCA1/2 mutation carriers? Am J Obstet Gynecol 204 (1): 19.e1-6, 2011.20619389
Dietl J, Wischhusen J, Häusler SF: The post-reproductive Fallopian tube: better removed? Hum Reprod 26 (11): 2918-24, 2011.21849300
Leblanc E, Narducci F, Farre I, et al.: Radical fimbriectomy: a reasonable temporary risk-reducing surgery for selected women with a germ line mutation of BRCA 1 or 2 genes? Rationale and preliminary development. Gynecol Oncol 121 (3): 472-6, 2011.21411127
Kwon JS, Tinker A, Pansegrau G, et al.: Prophylactic salpingectomy and delayed oophorectomy as an alternative for BRCA mutation carriers. Obstet Gynecol 121 (1): 14-24, 2013.23232752
Harmsen MG, IntHout J, Arts-de Jong M, et al.: Salpingectomy With Delayed Oophorectomy in BRCA1/2 Mutation Carriers: Estimating Ovarian Cancer Risk. Obstet Gynecol 127 (6): 1054-63, 2016.27159752
Nebgen DR, Hurteau J, Holman LL, et al.: Bilateral salpingectomy with delayed oophorectomy for ovarian cancer risk reduction: A pilot study in women with BRCA1/2 mutations. Gynecol Oncol 150 (1): 79-84, 2018.29735278
Steenbeek MP, Harmsen MG, Hoogerbrugge N, et al.: Association of Salpingectomy With Delayed Oophorectomy Versus Salpingo-oophorectomy With Quality of Life in BRCA1/2 Pathogenic Variant Carriers: A Nonrandomized Controlled Trial. JAMA Oncol 7 (8): 1203-1212, 2021.34081085
Evans DG, Gaarenstroom KN, Stirling D, et al.: Screening for familial ovarian cancer: poor survival of BRCA1/2 related cancers. J Med Genet 46 (9): 593-7, 2009.18413372
Rosenthal AN, Fraser L, Manchanda R, et al.: Results of annual screening in phase I of the United Kingdom familial ovarian cancer screening study highlight the need for strict adherence to screening schedule. J Clin Oncol 31 (1): 49-57, 2013.23213100
Skates SJ, Xu FJ, Yu YH, et al.: Toward an optimal algorithm for ovarian cancer screening with longitudinal tumor markers. Cancer 76 (10 Suppl): 2004-10, 1995.8634992
Skates SJ, Menon U, MacDonald N, et al.: Calculation of the risk of ovarian cancer from serial CA-125 values for preclinical detection in postmenopausal women. J Clin Oncol 21 (10 Suppl): 206s-210s, 2003.12743136
Menon U, Skates SJ, Lewis S, et al.: Prospective study using the risk of ovarian cancer algorithm to screen for ovarian cancer. J Clin Oncol 23 (31): 7919-26, 2005.16258091
Greene MH, Piedmonte M, Alberts D, et al.: A prospective study of risk-reducing salpingo-oophorectomy and longitudinal CA-125 screening among women at increased genetic risk of ovarian cancer: design and baseline characteristics: a Gynecologic Oncology Group study. Cancer Epidemiol Biomarkers Prev 17 (3): 594-604, 2008.18349277
Rebbeck TR, Friebel T, Wagner T, et al.: Effect of short-term hormone replacement therapy on breast cancer risk reduction after bilateral prophylactic oophorectomy in BRCA1 and BRCA2 mutation carriers: the PROSE Study Group. J Clin Oncol 23 (31): 7804-10, 2005.16219936
Eisen A, Lubinski J, Gronwald J, et al.: Hormone therapy and the risk of breast cancer in BRCA1 mutation carriers. J Natl Cancer Inst 100 (19): 1361-7, 2008.18812548
Kotsopoulos J, Huzarski T, Gronwald J, et al.: Hormone replacement therapy after menopause and risk of breast cancer in BRCA1 mutation carriers: a case-control study. Breast Cancer Res Treat 155 (2): 365-73, 2016.26780555
Chlebowski RT, Prentice RL: Menopausal hormone therapy in BRCA1 mutation carriers: uncertainty and caution. J Natl Cancer Inst 100 (19): 1341-3, 2008.18812547
Gao Y, Goldberg JE, Young TK, et al.: Breast Cancer Screening in High-Risk Men: A 12-year Longitudinal Observational Study of Male Breast Imaging Utilization and Outcomes. Radiology 293 (2): 282-291, 2019.31526252
Marino MA, Gucalp A, Leithner D, et al.: Mammographic screening in male patients at high risk for breast cancer: is it worth it? Breast Cancer Res Treat 177 (3): 705-711, 2019.31280425
Campos FAB, Rouleau E, Torrezan GT, et al.: Genetic Landscape of Male Breast Cancer. Cancers (Basel) 13 (14): , 2021.34298749
Fox S, Speirs V, Shaaban AM: Male breast cancer: an update. Virchows Arch 480 (1): 85-93, 2022.34458944
Hampel H, Bennett RL, Buchanan A, et al.: A practice guideline from the American College of Medical Genetics and Genomics and the National Society of Genetic Counselors: referral indications for cancer predisposition assessment. Genet Med 17 (1): 70-87, 2015.25394175
Bashford MT, Kohlman W, Everett J, et al.: Addendum: A practice guideline from the American College of Medical Genetics and Genomics and the National Society of Genetic Counselors: referral indications for cancer predisposition assessment. Genet Med 21 (12): 2844, 2019.31332281
Committee on Practice Bulletins–Gynecology, Committee on Genetics, Society of Gynecologic Oncology: Practice Bulletin No 182: Hereditary Breast and Ovarian Cancer Syndrome. Obstet Gynecol 130 (3): e110-e126, 2017.28832484
Robson ME, Bradbury AR, Arun B, et al.: American Society of Clinical Oncology Policy Statement Update: Genetic and Genomic Testing for Cancer Susceptibility. J Clin Oncol 33 (31): 3660-7, 2015.26324357
Sessa C, Balmaña J, Bober SL, et al.: Risk reduction and screening of cancer in hereditary breast-ovarian cancer syndromes: ESMO Clinical Practice Guideline. Ann Oncol 34 (1): 33-47, 2023.36307055
Berliner JL, Cummings SA, Boldt Burnett B, et al.: Risk assessment and genetic counseling for hereditary breast and ovarian cancer syndromes-Practice resource of the National Society of Genetic Counselors. J Genet Couns 30 (2): 342-360, 2021.33410258
Lancaster JM, Powell CB, Chen LM, et al.: Society of Gynecologic Oncology statement on risk assessment for inherited gynecologic cancer predispositions. Gynecol Oncol 136 (1): 3-7, 2015.25238946
Owens DK, Davidson KW, Krist AH, et al.: Risk Assessment, Genetic Counseling, and Genetic Testing for BRCA-Related Cancer: US Preventive Services Task Force Recommendation Statement. JAMA 322 (7): 652-665, 2019.31429903

## Cancer Treatment for BRCA1/2 Carriers

### Breast Cancer Treatment Strategies

#### Unique clinical and molecular features of BRCA1/2-associated breast cancers

BRCA1-associated breast cancers are more likely to be subtyped as triple negative (TNBC), (e.g., lacking hormone receptors [HRs] or human epidermal growth factor receptor 2 [HER2] receptors). BRCA2-associated breast cancers are more likely to be HR-positive, although TNBCs are overrepresented when compared with sporadic breast cancers.[1-3]

In translational studies of primary breast cancers, genes with the highest frequencies of somatic alterations in BRCA1/2-mutated breast cancers include TP53 and PIK3CA.[4] Microsatellite instability appears to be mutually exclusive to these cancers.[5]

Biomarkers relevant in cancer care, such as measures of homologous recombination deficiency (HRD) or tumor mutational burden, appear to be consistent across trajectory of BRCA1/2-associated breast cancers, although datasets are currently limited.[6]

#### Systemic therapy for BRCA1/2-related breast cancer

##### Chemotherapy

BRCA1/2-related breast cancers are currently treated with standard chemotherapy agents. Newer agents, such as lurbinectedin, are under investigation.[7]

An active question is the use of platinum chemotherapy for TNBCs in both the neoadjuvant and metastatic settings.

Multiple studies in the early-stage breast cancer setting have not shown a clear benefit of cisplatin for germline BRCA1/2 carriers.

- Fifty subjects with BRCA1/2 pathogenic variants participated in the GeparSixto trial (https://www.cancer.gov/clinicaltrials/NCT01426880). Adding platinum-based chemotherapy did not improve the pathological complete response (PCR) rate for these patients (interaction test: odds ratio [OR], 0.68; 95% confidence interval [CI], 0.17–2.68; P = .58).[8]
- The BrighTNess trial (https://www.cancer.gov/clinicaltrials/NCT02032277) matched subjects with germline BRCA1/2 pathogenic variants and early-stage TNBCs in a 1:2 ratio to controls with breast cancer and no BRCA1/2 variants to assess the benefit of platinum chemotherapy with a poly (ADP-ribose) polymerase (PARP) inhibitor (veliparib). PCR rates for BRCA1/2 carriers did not improve with carboplatin (OR, 0.24; 95% CI, 0.04–1.24; P = .09) or with a combination of carboplatin and veliparib (OR, 0.44; 95% CI, 0.10–1.84; P = .26).[9]
- A retrospective, real-world analysis of the Epidemiological Strategy and Medical Economics (ESME) cohort found that first-line, platinum-based chemotherapy was associated with better survival metrics when used prior to PARP inhibitors in 300 patients with germline BRCA1/2 variants.[10]
- One meta-analysis reported a difference in PCR rates among germline BRCA carriers in trials using cisplatin monotherapy and in trials using cisplatin combination therapies.[11]

In the metastatic breast cancer setting, the Triple Negative Breast Cancer Trial (TNT trial) compared carboplatin with docetaxel in 43 subjects with BRCA1/2 germline pathogenic variants. These patients had greater responses to carboplatin than to docetaxel (objective response rate [ORR], 68% in 17 of 25 carboplatin-treated subjects vs. 33.3% in 6 of 18 docetaxel-treated subjects; absolute difference, 34.7%; P = .03). The progression-free survival (PFS) was 6.8 months in participants who received carboplatin and 4.4 months in participants who received docetaxel (interaction test: P = .002). Overall survival (OS) values did not differ between the two groups.[12]

While the efficacy of platinum therapy is under investigation in this patient population, patients with BRCA1/2-associated breast cancers are more likely to receive platinum therapy from oncologists, per Surveillance, Epidemiology, and End Results (SEER) Program data.[13]

Chemotherapeutic toxicities are not known to be increased in BRCA1/2 carriers.[14] A real-world analysis of 543 BRCA1/2 carriers with breast cancer from the United States, Europe, and Israel found that nausea and neutropenia rates were similar in those who received platinum and nonplatinum-based chemotherapies.[15] However, rates of anemia increased in patients who received nonplatinum-based chemotherapy (nonplatinum-based chemotherapy, 38%; platinum-based chemotherapy, 20%).

Level of evidence: 1

##### Targeted therapy: PARP inhibitors for breast cancer

PARP inhibitors have demonstrated an OS benefit for patients with BRCA-related breast cancers in the adjuvant setting and a PFS benefit (but not OS) in the metastatic setting.[16]

Olaparib is approved by the U.S. Food and Drug Administration (FDA) for the adjuvant treatment of patients with high-risk TNBCs/HR-positive breast cancers and a germline BRCA1/2 pathogenic variant. This approval is based on the OlympiA trial (https://www.cancer.gov/clinicaltrials/NCT02032823): a randomized, placebo-controlled, phase III study of 1,836 patients with high-risk TNBCs/HR-positive breast cancers who completed neoadjuvant/adjuvant chemotherapy, surgery, and radiation therapies.[17] The primary end point of the trial was invasive disease-free survival (IDFS) after 3 years. IDFS occurred in 87.5% of participants in the olaparib group and 80.4% of participants in the placebo group (hazard ratio [HR] for distant disease or death, 0.57; 99.5% CI, 0.39–0.83; P < .001). In 2022, the OlympiA trial reported an OS benefit as well (HR, 0.68; 98.5% CI, 0.47–0.97; P = .009), with 4-year survival rates of 89.8% in the olaparib group and 86.4% in the placebo group.[18]

The FDA approved olaparib and talazoparib for the treatment of BRCA1/2-associated metastatic breast cancer. These approvals were granted based on the OlympiAD and EMBRACA trials:

- OlympiAD (https://www.cancer.gov/clinicaltrials/NCT02000622) (2017): Randomized phase III study of olaparib 302 patients with metastatic breast cancer. The control arm received the physician’s choice of chemotherapy (capecitabine, vinorelbine, or eribulin).[19] The primary end point of the trial was PFS, which was improved in patients who received olaparib (HR for disease progression or death, 0.58; 95% CI, 0.43–0.80; P < .001). In the 2019 follow-up study, the trial reported no significant differences in OS (HR, 0.90; 95% CI, 0.66–1.23; P = .513), although survival results were better in patients who did not receive chemotherapy.[20]
- EMBRACA (https://www.cancer.gov/clinicaltrials/NCT01945775) (2017): Randomized phase III study of talazoparib in 431 patients with metastatic breast cancer. The control arm received the physician’s choice of chemotherapy (capecitabine, eribulin, vinorelbine, or gemcitabine).[21] The primary endpoint of the trial was PFS, which improved in patients who received talazoparib (HR for disease progression or death, 0.54; 95% CI, 0.41–0.71; P < .001). In the 2020 follow-up study, the trial also reported no significant differences in OS (HR, 0.848; 95% CI, 0.67–1.073; P = .17).[22]

Veliparib demonstrated promising early results in this patient population in the phase III BROCADE3 study (https://www.cancer.gov/clinicaltrials/NCT02163694).[23,24] Pamiparib was also evaluated in a phase II study and showed initial promising results.[25] The BRAVO phase III study (https://www.cancer.gov/clinicaltrials/NCT01905592) of niraparib was terminated due to informative censoring in the control arm.[26]

Numerous clinical trials involving patients with both early and metastatic breast cancers are studying the use of PARP inhibitors in combination with other DNA damage repair agents, immunotherapies, and other targeted therapies to improve responses, as well as to broaden the patient population who may benefit.[27]

An active question is the risk of myelodysplastic syndrome (MDS)/acute leukemia associated with PARP inhibitor therapy. In a safety meta-analysis of randomized controlled trials using PARP inhibitor therapy (including the OlympiAD and EMBRACA trials), 5% of the treatment-related MDS/leukemia cases occurred in patients with breast cancer.[28] These results will likely evolve with further follow-up and more studies.

For more information about PARP inhibitor use in BRCA carriers with ovarian cancer, see the Systemic therapy with PARP inhibitors for ovarian cancer section.

Level of evidence: 1

##### Other targeted therapy

BRCA1/2-associated breast cancers are currently treated with standard targeted therapy agents.

Early studies suggest that patients who have germline BRCA1- and BRCA2-associated breast cancers may not respond as well to first-line cyclin-dependent kinase (CDK) 4/6 inhibitors that are given to individuals with metastatic breast cancers.[29] However, this remains an active area of research.

##### Immunotherapy

BRCA1/2-associated breast cancers are currently treated with immunotherapy, in accordance with the standard of care. However, it is unknown how best to integrate existing FDA approvals for immunotherapy in patients with TNBC who take PARP inhibitors and have germline BRCA1/2-associated breast cancers.[30]

Several small combination trials have been conducted in individuals with breast cancer. Although some patients respond to a combination of a PARP inhibitor and immunotherapy, conclusions regarding benefit are limited by nonrandomized designs and different PARP inhibitors/immunotherapy agents.[31-33]

The use of immunotherapy in patients with BRCA1/2 pathogenic variants and in combination with PARP inhibitors remains a major area of active research.[34]

Level of evidence: 2

#### Breast conservation and radiation therapy in BRCA1/2 carriers

While lumpectomy plus radiation therapy has become standard local-regional therapy for women with early-stage breast cancer, its use in women with a hereditary predisposition for breast cancer who do not choose immediate bilateral mastectomy is more complicated. Initial concerns about the potential for therapeutic radiation to induce tumors or cause excess toxicity in carriers of BRCA1/BRCA2 pathogenic variants were unfounded.[35 -38] Despite this, an increased rate of second primary breast cancer exists, which could impact treatment decisions.

Because of the established increased risk of second primary breast cancers, which may be up to 60% in younger women with BRCA1 pathogenic variants,[39] BRCA1/BRCA2 carriers frequently choose bilateral mastectomy at the time of their initial cancer diagnosis. For more information about genetic testing after a breast cancer diagnosis and uptake of risk-reducing mastectomy (RRM), see the Psychosocial Issues in Hereditary Breast and Gynecologic Cancers section in Genetics of Breast and Gynecologic Cancers. However, several studies support the use of breast conservation therapy as a reasonable option to treat the primary tumor.[40-42] The risk of ipsilateral recurrence at 10 years has been estimated to be between 10% to 15% and is similar to that seen in noncarriers.[39-43] Studies with longer periods of follow-up demonstrate risks of ipsilateral breast events at 15 years to be as high as 24%, largely resulting from ipsilateral second breast cancers (rather than relapse of the primary tumor).[40 ,42,44] In a study of 1,947 consecutive Chinese women treated with breast conservation for primary breast cancer (103 with pathogenic variants in BRCA1/BRCA2 and 1,844 noncarriers), the rate of ipsilateral breast tumor development (new primary or recurrent disease) was 3.9% in pathogenic variant carriers and 2% in noncarriers (P = .16). In these cases, however, the new primary rate was significantly higher in those with a pathogenic variant compared with noncarriers (3.9% vs. 0.6%, respectively; P < .01).[44] Although not entirely consistent across studies, radiation therapy, chemotherapy, oophorectomy, and tamoxifen are associated with a decreased risk of ipsilateral events,[40-43] as is the case in sporadic breast cancer. The risk of contralateral breast cancer (CBC) does not appear to differ in women undergoing breast conservation therapy versus unilateral mastectomy, suggesting no added risk of CBC from scattered radiation.[40] This finding is supported by a population-based case-control study of women diagnosed with breast cancer before the age of 55 years.[45] All women were genotyped for BRCA1/BRCA2. Although there was a significant fourfold risk of CBC in carriers compared with noncarriers, carriers who were exposed to radiation therapy for the first primary were not at increased risk of CBC compared with carriers who were not exposed. (Refer to the Mammography section for more information about radiation and breast cancer risk.) Finally, no difference in OS at 15 years has been seen between carriers of BRCA1/BRCA2 pathogenic variants choosing breast conservation therapy and carriers choosing mastectomy.[40]

Level of evidence: 3a

### Ovarian Cancer Treatment Strategies

The molecular mechanisms that explain the improved prognosis in hereditary BRCA-associated ovarian cancers are unknown but may be related to the function of BRCA genes. BRCA genes play an important role in cell-cycle checkpoint activation and in the repair of damaged DNA via homologous recombination.[46,47] In addition to BRCA, other genes maintain homologous recombination, such as ATM, BARD1, PALB2, BRIP1, RAD51, BLM, CHEK2, and NBN. Comprehensive genetic testing of larger numbers of ovarian cancers has shown that approximately 50% of serous ovarian tumors may have somatic variants or germline variants leading to a defective homologous recombination.[48]

Deficiencies in homologous repair can impair the cells’ ability to repair DNA cross-links that result from certain chemotherapy agents, such as cisplatin. Preclinical data has demonstrated BRCA1 impacts chemosensitivity in breast cancer and ovarian cancer cell lines. Reduced BRCA1 protein expression has been shown to enhance cisplatin chemosensitivity.[49] Patients with BRCA-associated ovarian cancer have shown improved responses to both first-line and subsequent platinum-based chemotherapy compared with patients with sporadic cancers, which may contribute to their better outcome.[50,51] Women with ovarian cancer whose tumors have HRD, resulting from either germline variants or somatic variants, have improved survival compared with women with an intact homologous recombination. Most homologous recombination repair gene variants consist of somatic variants or germline variants in BRCA1 and BRCA2, with one-third contributed by variants in other homologous repair genes.[52,53]

PARP pathway inhibitors have been studied for the treatment of BRCA1- or BRCA2-deficient ovarian cancers. (Refer to the Systemic therapy with PARP inhibitors for ovarian cancer section for more information about PARP inhibitors.) While PARP is involved in the repair of single-stranded breaks by base excision repair, BRCA1 and BRCA2 are active in the repair of double-stranded DNA breaks by homologous recombination. Therefore, it was hypothesized that inhibiting base excision repair with PARP inhibition in BRCA1- or BRCA2-deficient tumors leads to enhanced cell death, as two separate repair mechanisms would be compromised—the concept of synthetic lethality. The same concept may apply to tumors with HRD, and consequently, PARP inhibitors may have expanded use in women whose tumors have any homologous recombination defects beyond pathogenic variants in BRCA genes. In clinical practice, there are different tumor assays available to determine HRD tumors, which vary by method and definition. More study of PARP inhibitors in HRD ovarian cancers is ongoing.

#### Systemic therapy with PARP inhibitors for ovarian cancer

##### Olaparib

Studies have used PARP inhibitors in ovarian cancer after platinum-based chemotherapy. A phase I study of olaparib, an oral PARP inhibitor, demonstrated tolerability and activity in carriers of BRCA1 and BRCA2 pathogenic variants with ovarian, breast, and prostate cancers.[54] A phase II trial of two different doses of olaparib demonstrated tolerability and efficacy in patients with recurrent ovarian cancer and BRCA1 or BRCA2 pathogenic variants.[55] The overall response rate was 33% (11 of 33 patients) in the cohort receiving 400 mg twice daily and 13% (3 of 24 patients) in the cohort receiving 100 mg twice daily (i.e., 16 capsules daily). The most frequent side effects were mild nausea and fatigue.[56] In addition to patients with germline BRCA1 or BRCA2 pathogenic variants, PARP inhibitors also may be useful in patients with ovarian cancer and somatic BRCA1 or BRCA2 mutations or with epigenetic silencing of the genes.[57]

Several phase II treatment studies have explored the efficacy of olaparib in patients with recurrent ovarian cancer, in both platinum-sensitive and platinum-resistant disease. Olaparib at 400 mg twice daily was used in a single-arm study to treat a spectrum of 298 BRCA-associated cancers, including breast, pancreas, prostate, and ovarian. Of the 193 women with ovarian cancer treated with olaparib, 31% had a response, and 40.4% had stable disease that persisted for at least 8 weeks.[58] Among the 154 women previously treated with at least three lines of chemotherapy, a similar overall response rate of 30% was seen, with comparable median durations of response of 8.2 months for platinum-sensitive disease and 8.0 months for platinum-resistant disease.[59] Another study of 173 patients with platinum-sensitive disease were treated with paclitaxel/carboplatin plus olaparib versus paclitaxel/carboplatin alone. The PFS was significantly longer in the olaparib group than the control group (12.2 vs. 9.6 months) (HR, 0.51; 95% CI, 0.34–0.77), especially in the subgroup of patients with BRCA pathogenic variants (HR, 0.21; 95% CI, 0.08–0.55). There were no differences in OS between the olaparib and control groups.[60]

In contrast, other studies found that BRCA status did not predict survival advantage in women with platinum-sensitive ovarian cancer treated with olaparib. A randomized open-label trial assigned 90 women with recurrent platinum-sensitive ovarian cancer to either olaparib or cediranib and olaparib. Median PFS was significantly longer with the combination (17.7 mo vs. 9 mo) (HR, 0.42; 95% CI, 0.23–0.76). Subset analysis showed that combination cediranib and olaparib resulted in significantly longer PFS in the 43 BRCA wild-type/unknown patients than did single agent olaparib (16.5 mo vs. 5.7 mo) (HR, 0.32; P = .008) and a smaller trend toward increased PFS in 47 women with BRCA pathogenic variants (19.4 mo vs. 16.5 mo) (HR, 0.55; P = .16).[61]

In another study, women with BRCA1/BRCA2 pathogenic variants and recurrent ovarian cancer within 12 months of a prior platinum-based regimen were randomly assigned to receive doxorubicin hydrochloride liposome (Doxil) (n = 33) versus olaparib at 200 mg twice daily (n = 32) versus olaparib at 400 mg twice daily (n = 32). This study did not show a difference in PFS between the groups, which was the primary endpoint.[62] Of interest, the doxorubicin hydrochloride liposome arm had a higher response rate than anticipated, consistent with other studies demonstrating that BRCA1/BRCA2-associated ovarian cancers may be more sensitive to this drug than sporadic ovarian cancers are.[63,64] Another study demonstrated significant responses to olaparib in patients with recurrent ovarian cancer, including patients with a BRCA1/BRCA2 pathogenic variant (ORR, 41%) and patients without a BRCA1/BRCA2 pathogenic variant (ORR, 24%).[65] This study emphasizes that certain sporadic ovarian cancers, particularly those of high-grade serous histology, may have properties similar to tumors related to a BRCA1/BRCA2 pathogenic variant.

As maintenance treatment, olaparib has shown significantly improved PFS in platinum-sensitive recurrent ovarian cancer. In a randomized controlled study of 265 patients (Study 19 (https://www.cancer.gov/clinicaltrials/NCT00753545)), those who received olaparib had a PFS of 8.4 months compared with 4.8 months in those who received the placebo (HR, 0.35; 95% CI, 0.25–0.49).[66] Within the cohort, the 136 patients with BRCA pathogenic variants demonstrated the most benefit with olaparib compared with placebo, with a PFS of 11.2 versus 4.3 months (HR, 0.18; 95% CI, 0.1–0.31).[67] There was no OS difference observed in the entire cohort, or in the carriers of BRCA pathogenic variants. A subsequent post hoc exploratory analysis excluded patients with BRCA pathogenic variants who received a PARP inhibitor at the time of progression to minimize the confounding influence on OS. In this group of 97 patients, an improved OS HR of 0.52 (95% CI, 0.28–0.97) was associated with olaparib, compared with placebo.[68] The more mature Study 19 data, after more than 5 years of follow-up, showed a trend towards OS benefit but did not meet the a priori significance threshold of P < .0001 with olaparib compared with placebo in the entire cohort (29.8 mo vs. 27.8 mo; HR, 0.73; 95% CI, 0.55–0.96), or among BRCA pathogenic variant carriers treated with olaparib (24.5 mo vs. 26.6 mo; HR, 0.62; 95% CI, 0.41–0.94).[69] Olaparib tablets have been shown to be effective maintenance therapy, compared with placebo, in a similar population of women with recurrent, platinum-sensitive ovarian cancer and BRCA pathogenic variants (SOLO2 trial (https://www.cancer.gov/clinicaltrials/NCT01874353)). Olaparib resulted in a median PFS of 19.1 months versus 5.5 months for placebo (HR, 0.30; 95% CI, 0.22–0.41). Olaparib tablets offer the advantage of a reduced daily pill burden (two tablets twice daily) compared with 16 capsules daily.[70]

Olaparib has demonstrated significant benefit as maintenance treatment in women with newly diagnosed advanced-stage, BRCA-associated ovarian cancer following response to primary treatment. The SOLO-1 (https://www.cancer.gov/clinicaltrials/NCT01844986) trial randomly assigned 391 women with BRCA pathogenic variants to receive either olaparib 300 mg twice daily (n = 260) or placebo (n = 131) for 2 years after their primary surgeries and platinum-based chemotherapy. After a median follow-up of 41 months, women receiving olaparib had a 70% lower risk of disease progression or death compared with women receiving placebo with an estimated improved PFS of approximately 3 years.[71] Within 3 years, disease progression or death occurred in 102 of 260 women (39%) in the olaparib group and 96 of 131 women (73%) in the placebo group. There was a durable survival benefit for up to 5 years of follow-up.[72] Side effects resulted in a dose reduction in 28% of patients and dose interruptions in more than half of patients. Fatigue and nausea were common side effects and reasons for dose reductions.

##### Rucaparib

Rucaparib is a small molecule inhibitor of PARP-1, -2, and -3 and was approved in the United States for the treatment of advanced germline BRCA1/BRCA2-associated ovarian cancer in December 2016. A phase II study found that continuous dosing provided better response rates than intermittent dosing in women with pathogenic BRCA-associated breast and ovarian cancer.[73] A subsequent phase I/II dose-finding study selected a dose of 600 mg twice daily on the basis of manageable toxicity and a response rate of 59.5% in 42 women with recurrent, germline BRCA-associated, high-grade serous cancer who had received between two and four prior treatment regimens. Common grade 3 toxicities included fatigue, nausea, and anemia.[74]

The ARIEL-2 (https://www.cancer.gov/clinicaltrials/NCT01891344) phase II study found that rucaparib was effective in the treatment of recurrent, high-grade, platinum-sensitive ovarian cancer in women with BRCA variants, but also in BRCA wild-type women with high genomic loss of heterozygosity (LOH), which is a likely marker of HRD cancers. The study enrolled 206 women, of whom 40 had germline pathogenic variants or somatic variants in BRCA. An additional 82 were BRCA wild-type but had high LOH. Median PFS was significantly longer in the BRCA variant subgroup (12.8 mo) (HR, 0.27; 95% CI, 0.16–44), and the high LOH subgroup (5.8 mo) (HR, 0.62; 95% CI, 0.42–0.90), compared with the low LOH subgroup (5.2 mo). The authors concluded that both BRCA variant status and LOH score, as a surrogate for HRD, were molecular predictors of rucaparib sensitivity in women with recurrent, platinum-sensitive, high-grade ovarian cancer.[75]

A phase III trial assessed rucaparib versus placebo in 576 women with recurrent, platinum-sensitive, high-grade ovarian cancer after response to second line, or greater, platinum chemotherapy. The study found that 196 women had BRCA pathogenic variants: 130 germline variants and 56 somatic variants. Median PFS of women in the rucaparib group was 10.8 versus 5.4 months (HR, 0.35; 95% CI, 0.30–0.45). Median PFS was the most prolonged in BRCA-associated ovarian cancer: 16.6 months in the rucaparib group versus 5.4 months in the placebo group (HR, 0.23; 95% CI, 0.16–0.34). In women with HRD cancers, the median PFS was 13.6 versus 5.4 months (HR, 0.32; 95% CI, 0.24–0.42). On the basis of these data, the authors concluded that platinum sensitivity alone was a sufficient marker to predict benefit from rucaparib in women with advanced high-grade ovarian cancer, without requiring additional HRD or BRCA testing.[76]

##### Niraparib

Niraparib is a selective inhibitor of PARP-1 and -2. A phase I dose-finding study observed a response rate of 42% with 300 mg daily in women with recurrent, BRCA-associated solid tumors.[77] In a cohort of 500 patients with platinum-sensitive, recurrent ovarian cancer, 234 received niraparib maintenance treatment and 116 received placebo (NOVA trial (https://www.cancer.gov/clinicaltrials/NCT01847274)).[78] Niraparib maintenance resulted in improved PFS in BRCA pathogenic variant carriers (at 21 mo) and in wild-type patients with HRD positivity (at 12 mo) compared with wild-type patients without HRD tumor positivity (at 9 mo). Consistent with prior data, patients with germline BRCA pathogenic variants had the longest PFS of the three groups. Based upon the broad activity of niraparib maintenance in heavily pretreated women with ovarian cancer, regardless of platinum response or variant status, the QUADRA (https://www.cancer.gov/clinicaltrials/NCT02354586) phase II trial studied the antitumor activity of niraparib in 463 women with recurrent, measurable ovarian cancer. Women had received a median of four prior lines of treatment. Twenty-eight percent of women had an overall response with a median duration of 9 months, which was improved in platinum sensitive, HRD-positive women.[79]

More mature data are necessary to determine whether platinum sensitivity alone is a marker of response to PARP inhibitors in women with BRCA pathogenic variants, and the optimal timing of PARP inhibitors as treatment or as maintenance therapy. HRD status may also be used to predict response to PARP treatment on the basis of a better understanding of the multiple genes involved in homologous repair pathways.

Level of evidence: 3dii

### Treatment Strategies for Prostate Cancer

For more information on treating BRCA1/BRCA2 carriers diagnosed with prostate cancer, see the BRCA1 and BRCA2 and the Impact of Germline Genetics on Management and Treatment of Metastatic Prostate Cancer sections in Genetics of Prostate Cancer.

### References

Mavaddat N, Dorling L, Carvalho S, et al.: Pathology of Tumors Associated With Pathogenic Germline Variants in 9 Breast Cancer Susceptibility Genes. JAMA Oncol 8 (3): e216744, 2022.35084436
Atchley DP, Albarracin CT, Lopez A, et al.: Clinical and pathologic characteristics of patients with BRCA-positive and BRCA-negative breast cancer. J Clin Oncol 26 (26): 4282-8, 2008.18779615
Lambertini M, Ceppi M, Hamy AS, et al.: Clinical behavior and outcomes of breast cancer in young women with germline BRCA pathogenic variants. NPJ Breast Cancer 7 (1): 16, 2021.33579978
Inagaki-Kawata Y, Yoshida K, Kawaguchi-Sakita N, et al.: Genetic and clinical landscape of breast cancers with germline BRCA1/2 variants. Commun Biol 3 (1): 578, 2020.33067557
Sokol ES, Jin DX, Fine A, et al.: PARP Inhibitor Insensitivity to BRCA1/2 Monoallelic Mutations in Microsatellite Instability-High Cancers. JCO Precis Oncol 6: e2100531, 2022.35772050
Shah JB, Pueschl D, Wubbenhorst B, et al.: Analysis of matched primary and recurrent BRCA1/2 mutation-associated tumors identifies recurrence-specific drivers. Nat Commun 13 (1): 6728, 2022.36344544
Boni V, Pistilli B, Braña I, et al.: Lurbinectedin, a selective inhibitor of oncogenic transcription, in patients with pretreated germline BRCA1/2 metastatic breast cancer: results from a phase II basket study. ESMO Open 7 (5): 100571, 2022.36037567
Hahnen E, Lederer B, Hauke J, et al.: Germline Mutation Status, Pathological Complete Response, and Disease-Free Survival in Triple-Negative Breast Cancer: Secondary Analysis of the GeparSixto Randomized Clinical Trial. JAMA Oncol 3 (10): 1378-1385, 2017.28715532
Metzger-Filho O, Collier K, Asad S, et al.: Matched cohort study of germline BRCA mutation carriers with triple negative breast cancer in brightness. NPJ Breast Cancer 7 (1): 142, 2021.34764307
Jacot W, Lusque A, Vicier C, et al.: Outcomes of patients with HER2-negative metastatic breast cancer after platinum- and non-platinum-based first-line chemotherapy among patients with and without pathogenic germline BRCA1/2 mutations. Br J Cancer 127 (11): 1963-1973, 2022.36207609
Caramelo O, Silva C, Caramelo F, et al.: Efficacy of different neoadjuvant treatment regimens in BRCA-mutated triple negative breast cancer: a systematic review and meta-analysis. Hered Cancer Clin Pract 20 (1): 34, 2022.36085046
Tutt A, Tovey H, Cheang MCU, et al.: Carboplatin in BRCA1/2-mutated and triple-negative breast cancer BRCAness subgroups: the TNT Trial. Nat Med 24 (5): 628-637, 2018.29713086
Kurian AW, Abrahamse P, Hamilton AS, et al.: Chemotherapy Regimens Received by Women With BRCA1/2 Pathogenic Variants for Early Stage Breast Cancer Treatment. JNCI Cancer Spectr 6 (4): , 2022.35723570
Bayraktar S, Zhou JZ, Bassett R, et al.: Clinical outcome and toxicity from taxanes in breast cancer patients with BRCA1 and BRCA2 pathogenic germline mutations. Breast J 26 (8): 1572-1582, 2020.32497289
Mahtani R, Niyazov A, Arondekar B, et al.: Real-world study of patients with germline BRCA1/2-mutated human epidermal growth factor receptor 2‒Negative advanced breast cancer: Patient demographics, treatment patterns, adverse events, and physician-reported satisfaction in the United States, Europe, and Israel. Breast 66: 236-244, 2022.36368161
Henry NL, Somerfield MR, Dayao Z, et al.: Biomarkers for Systemic Therapy in Metastatic Breast Cancer: ASCO Guideline Update. J Clin Oncol 40 (27): 3205-3221, 2022.35759724
Tutt ANJ, Garber JE, Kaufman B, et al.: Adjuvant Olaparib for Patients with BRCA1- or BRCA2-Mutated Breast Cancer. N Engl J Med 384 (25): 2394-2405, 2021.34081848
Geyer CE, Garber JE, Gelber RD, et al.: Overall survival in the OlympiA phase III trial of adjuvant olaparib in patients with germline pathogenic variants in BRCA1/2 and high-risk, early breast cancer. Ann Oncol 33 (12): 1250-1268, 2022.36228963
Robson M, Im SA, Senkus E, et al.: Olaparib for Metastatic Breast Cancer in Patients with a Germline BRCA Mutation. N Engl J Med 377 (6): 523-533, 2017.28578601
Robson ME, Tung N, Conte P, et al.: OlympiAD final overall survival and tolerability results: Olaparib versus chemotherapy treatment of physician's choice in patients with a germline BRCA mutation and HER2-negative metastatic breast cancer. Ann Oncol 30 (4): 558-566, 2019.30689707
Litton JK, Rugo HS, Ettl J, et al.: Talazoparib in Patients with Advanced Breast Cancer and a Germline BRCA Mutation. N Engl J Med 379 (8): 753-763, 2018.30110579
Litton JK, Hurvitz SA, Mina LA, et al.: Talazoparib versus chemotherapy in patients with germline BRCA1/2-mutated HER2-negative advanced breast cancer: final overall survival results from the EMBRACA trial. Ann Oncol 31 (11): 1526-1535, 2020.32828825
Han HS, Arun BK, Kaufman B, et al.: Veliparib monotherapy following carboplatin/paclitaxel plus veliparib combination therapy in patients with germline BRCA-associated advanced breast cancer: results of exploratory analyses from the phase III BROCADE3 trial. Ann Oncol 33 (3): 299-309, 2022.34861374
Arun BK, Han HS, Kaufman B, et al.: Efficacy and safety of first-line veliparib and carboplatin-paclitaxel in patients with HER2- advanced germline BRCA+ breast cancer: Subgroup analysis of a randomised clinical trial. Eur J Cancer 154: 35-45, 2021.34243076
Xu B, Sun T, Shi Y, et al.: Pamiparib in patients with locally advanced or metastatic HER2-negative breast cancer with germline BRCA mutations: a phase II study. Breast Cancer Res Treat 197 (3): 489-501, 2023.36459284
Turner NC, Balmaña J, Poncet C, et al.: Niraparib for Advanced Breast Cancer with Germline BRCA1 and BRCA2 Mutations: the EORTC 1307-BCG/BIG5-13/TESARO PR-30-50-10-C BRAVO Study. Clin Cancer Res 27 (20): 5482-5491, 2021.34301749
Kammula AV, Schäffer AA, Rajagopal PS: Characterization of Oncology Clinical Trials Using Germline Genetic Data. JAMA Netw Open 5 (11): e2242370, 2022.36383380
Morice PM, Leary A, Dolladille C, et al.: Myelodysplastic syndrome and acute myeloid leukaemia in patients treated with PARP inhibitors: a safety meta-analysis of randomised controlled trials and a retrospective study of the WHO pharmacovigilance database. Lancet Haematol 8 (2): e122-e134, 2021.33347814
Collins JM, Nordstrom BL, McLaurin KK, et al.: A Real-World Evidence Study of CDK4/6 Inhibitor Treatment Patterns and Outcomes in Metastatic Breast Cancer by Germline BRCA Mutation Status. Oncol Ther 9 (2): 575-589, 2021.34308518
Desai NV, Zakalik D, Somerfield MR, et al.: Q and A: A New Standard of Care for Germline BRCA1 and/or BRCA2 Mutation Carriers With Early-Stage Breast Cancer. JCO Oncol Pract 18 (6): 427-429, 2022.34995080
Vinayak S, Tolaney SM, Schwartzberg L, et al.: Open-label Clinical Trial of Niraparib Combined With Pembrolizumab for Treatment of Advanced or Metastatic Triple-Negative Breast Cancer. JAMA Oncol 5 (8): 1132-1140, 2019.31194225
Domchek SM, Postel-Vinay S, Im SA, et al.: Olaparib and durvalumab in patients with germline BRCA-mutated metastatic breast cancer (MEDIOLA): an open-label, multicentre, phase 1/2, basket study. Lancet Oncol 21 (9): 1155-1164, 2020.32771088
Schram AM, Colombo N, Arrowsmith E, et al.: Avelumab Plus Talazoparib in Patients With BRCA1/2- or ATM-Altered Advanced Solid Tumors: Results From JAVELIN BRCA/ATM, an Open-Label, Multicenter, Phase 2b, Tumor-Agnostic Trial. JAMA Oncol 9 (1): 29-39, 2023.36394867
Gupta T, Vinayak S, Telli M: Emerging strategies: PARP inhibitors in combination with immune checkpoint blockade in BRCA1 and BRCA2 mutation-associated and triple-negative breast cancer. Breast Cancer Res Treat 197 (1): 51-56, 2023.36318381
Leong T, Whitty J, Keilar M, et al.: Mutation analysis of BRCA1 and BRCA2 cancer predisposition genes in radiation hypersensitive cancer patients. Int J Radiat Oncol Biol Phys 48 (4): 959-65, 2000.11072151
Pierce LJ, Strawderman M, Narod SA, et al.: Effect of radiotherapy after breast-conserving treatment in women with breast cancer and germline BRCA1/2 mutations. J Clin Oncol 18 (19): 3360-9, 2000.11013276 20469577
Shanley S, McReynolds K, Ardern-Jones A, et al.: Late toxicity is not increased in BRCA1/BRCA2 mutation carriers undergoing breast radiotherapy in the United Kingdom. Clin Cancer Res 12 (23): 7025-32, 2006.17145824
Goel V, Sharma D, Sharma A, et al.: A systematic review exploring the role of modern radiation for the treatment of Hereditary or Familial Breast Cancer. Radiother Oncol 176: 59-67, 2022.36184999
Graeser MK, Engel C, Rhiem K, et al.: Contralateral breast cancer risk in BRCA1 and BRCA2 mutation carriers. J Clin Oncol 27 (35): 5887-92, 2009.19858402
Pierce LJ, Phillips KA, Griffith KA, et al.: Local therapy in BRCA1 and BRCA2 mutation carriers with operable breast cancer: comparison of breast conservation and mastectomy. Breast Cancer Res Treat 121 (2): 389-98, 2010.20411323
Kirova YM, Savignoni A, Sigal-Zafrani B, et al.: Is the breast-conserving treatment with radiotherapy appropriate in BRCA1/2 mutation carriers? Long-term results and review of the literature. Breast Cancer Res Treat 120 (1): 119-26, 2010.20033769
Metcalfe K, Lynch HT, Ghadirian P, et al.: Risk of ipsilateral breast cancer in BRCA1 and BRCA2 mutation carriers. Breast Cancer Res Treat 127 (1): 287-96, 2011.21221768
Reding KW, Bernstein JL, Langholz BM, et al.: Adjuvant systemic therapy for breast cancer in BRCA1/BRCA2 mutation carriers in a population-based study of risk of contralateral breast cancer. Breast Cancer Res Treat 123 (2): 491-8, 2010.20135344
Cao W, Xie Y, He Y, et al.: Risk of ipsilateral breast tumor recurrence in primary invasive breast cancer following breast-conserving surgery with BRCA1 and BRCA2 mutation in China. Breast Cancer Res Treat 175 (3): 749-754, 2019.30895535
Bernstein JL, Thomas DC, Shore RE, et al.: Contralateral breast cancer after radiotherapy among BRCA1 and BRCA2 mutation carriers: a WECARE study report. Eur J Cancer 49 (14): 2979-85, 2013.23706288
Yang H, Jeffrey PD, Miller J, et al.: BRCA2 function in DNA binding and recombination from a BRCA2-DSS1-ssDNA structure. Science 297 (5588): 1837-48, 2002.12228710 22216021
Xu X, Weaver Z, Linke SP, et al.: Centrosome amplification and a defective G2-M cell cycle checkpoint induce genetic instability in BRCA1 exon 11 isoform-deficient cells. Mol Cell 3 (3): 389-95, 1999.10198641
Cancer Genome Atlas Research Network: Integrated genomic analyses of ovarian carcinoma. Nature 474 (7353): 609-15, 2011.21720365
Husain A, He G, Venkatraman ES, et al.: BRCA1 up-regulation is associated with repair-mediated resistance to cis-diamminedichloroplatinum(II). Cancer Res 58 (6): 1120-3, 1998.9515792
Tan DS, Rothermundt C, Thomas K, et al.: "BRCAness" syndrome in ovarian cancer: a case-control study describing the clinical features and outcome of patients with epithelial ovarian cancer associated with BRCA1 and BRCA2 mutations. J Clin Oncol 26 (34): 5530-6, 2008.18955455
Cass I, Baldwin RL, Varkey T, et al.: Improved survival in women with BRCA-associated ovarian carcinoma. Cancer 97 (9): 2187-95, 2003.12712470 22597306
Pennington KP, Walsh T, Harrell MI, et al.: Germline and somatic mutations in homologous recombination genes predict platinum response and survival in ovarian, fallopian tube, and peritoneal carcinomas. Clin Cancer Res 20 (3): 764-75, 2014.24240112
Norquist BM, Brady MF, Harrell MI, et al.: Mutations in Homologous Recombination Genes and Outcomes in Ovarian Carcinoma Patients in GOG 218: An NRG Oncology/Gynecologic Oncology Group Study. Clin Cancer Res 24 (4): 777-783, 2018.29191972
Fong PC, Boss DS, Yap TA, et al.: Inhibition of poly(ADP-ribose) polymerase in tumors from BRCA mutation carriers. N Engl J Med 361 (2): 123-34, 2009.19553641
Audeh MW, Carmichael J, Penson RT, et al.: Oral poly(ADP-ribose) polymerase inhibitor olaparib in patients with BRCA1 or BRCA2 mutations and recurrent ovarian cancer: a proof-of-concept trial. Lancet 376 (9737): 245-51, 2010.20609468
Fong PC, Yap TA, Boss DS, et al.: Poly(ADP)-ribose polymerase inhibition: frequent durable responses in BRCA carrier ovarian cancer correlating with platinum-free interval. J Clin Oncol 28 (15): 2512-9, 2010.20406929
Hennessy BT, Timms KM, Carey MS, et al.: Somatic mutations in BRCA1 and BRCA2 could expand the number of patients that benefit from poly (ADP ribose) polymerase inhibitors in ovarian cancer. J Clin Oncol 28 (22): 3570-6, 2010.20606085
Kaufman B, Shapira-Frommer R, Schmutzler RK, et al.: Olaparib monotherapy in patients with advanced cancer and a germline BRCA1/2 mutation. J Clin Oncol 33 (3): 244-50, 2015.25366685
Domchek SM, Aghajanian C, Shapira-Frommer R, et al.: Efficacy and safety of olaparib monotherapy in germline BRCA1/2 mutation carriers with advanced ovarian cancer and three or more lines of prior therapy. Gynecol Oncol 140 (2): 199-203, 2016.26723501
Oza AM, Cibula D, Benzaquen AO, et al.: Olaparib combined with chemotherapy for recurrent platinum-sensitive ovarian cancer: a randomised phase 2 trial. Lancet Oncol 16 (1): 87-97, 2015.25481791
Liu JF, Barry WT, Birrer M, et al.: Combination cediranib and olaparib versus olaparib alone for women with recurrent platinum-sensitive ovarian cancer: a randomised phase 2 study. Lancet Oncol 15 (11): 1207-14, 2014.25218906
Kaye SB, Lubinski J, Matulonis U, et al.: Phase II, open-label, randomized, multicenter study comparing the efficacy and safety of olaparib, a poly (ADP-ribose) polymerase inhibitor, and pegylated liposomal doxorubicin in patients with BRCA1 or BRCA2 mutations and recurrent ovarian cancer. J Clin Oncol 30 (4): 372-9, 2012.22203755
Adams SF, Marsh EB, Elmasri W, et al.: A high response rate to liposomal doxorubicin is seen among women with BRCA mutations treated for recurrent epithelial ovarian cancer. Gynecol Oncol 123 (3): 486-91, 2011.21945552
Safra T, Borgato L, Nicoletto MO, et al.: BRCA mutation status and determinant of outcome in women with recurrent epithelial ovarian cancer treated with pegylated liposomal doxorubicin. Mol Cancer Ther 10 (10): 2000-7, 2011.21835933
Gelmon KA, Tischkowitz M, Mackay H, et al.: Olaparib in patients with recurrent high-grade serous or poorly differentiated ovarian carcinoma or triple-negative breast cancer: a phase 2, multicentre, open-label, non-randomised study. Lancet Oncol 12 (9): 852-61, 2011.21862407
Ledermann J, Harter P, Gourley C, et al.: Olaparib maintenance therapy in platinum-sensitive relapsed ovarian cancer. N Engl J Med 366 (15): 1382-92, 2012.22452356
Ledermann J, Harter P, Gourley C, et al.: Olaparib maintenance therapy in patients with platinum-sensitive relapsed serous ovarian cancer: a preplanned retrospective analysis of outcomes by BRCA status in a randomised phase 2 trial. Lancet Oncol 15 (8): 852-61, 2014.24882434
Matulonis UA, Harter P, Gourley C, et al.: Olaparib maintenance therapy in patients with platinum-sensitive, relapsed serous ovarian cancer and a BRCA mutation: Overall survival adjusted for postprogression poly(adenosine diphosphate ribose) polymerase inhibitor therapy. Cancer 122 (12): 1844-52, 2016.27062051
Ledermann JA, Harter P, Gourley C, et al.: Overall survival in patients with platinum-sensitive recurrent serous ovarian cancer receiving olaparib maintenance monotherapy: an updated analysis from a randomised, placebo-controlled, double-blind, phase 2 trial. Lancet Oncol 17 (11): 1579-1589, 2016.27617661
Pujade-Lauraine E, Ledermann JA, Selle F, et al.: Olaparib tablets as maintenance therapy in patients with platinum-sensitive, relapsed ovarian cancer and a BRCA1/2 mutation (SOLO2/ENGOT-Ov21): a double-blind, randomised, placebo-controlled, phase 3 trial. Lancet Oncol 18 (9): 1274-1284, 2017.28754483
Moore K, Colombo N, Scambia G, et al.: Maintenance Olaparib in Patients with Newly Diagnosed Advanced Ovarian Cancer. N Engl J Med 379 (26): 2495-2505, 2018.30345884
Banerjee S, Moore KN, Colombo N, et al.: Maintenance olaparib for patients with newly diagnosed advanced ovarian cancer and a BRCA mutation (SOLO1/GOG 3004): 5-year follow-up of a randomised, double-blind, placebo-controlled, phase 3 trial. Lancet Oncol 22 (12): 1721-1731, 2021.34715071
Drew Y, Ledermann J, Hall G, et al.: Phase 2 multicentre trial investigating intermittent and continuous dosing schedules of the poly(ADP-ribose) polymerase inhibitor rucaparib in germline BRCA mutation carriers with advanced ovarian and breast cancer. Br J Cancer 114 (7): 723-30, 2016.27002934
Kristeleit R, Shapiro GI, Burris HA, et al.: A Phase I-II Study of the Oral PARP Inhibitor Rucaparib in Patients with Germline BRCA1/2-Mutated Ovarian Carcinoma or Other Solid Tumors. Clin Cancer Res 23 (15): 4095-4106, 2017.28264872
Swisher EM, Lin KK, Oza AM, et al.: Rucaparib in relapsed, platinum-sensitive high-grade ovarian carcinoma (ARIEL2 Part 1): an international, multicentre, open-label, phase 2 trial. Lancet Oncol 18 (1): 75-87, 2017.27908594
Coleman RL, Oza AM, Lorusso D, et al.: Rucaparib maintenance treatment for recurrent ovarian carcinoma after response to platinum therapy (ARIEL3): a randomised, double-blind, placebo-controlled, phase 3 trial. Lancet 390 (10106): 1949-1961, 2017.28916367
Sandhu SK, Schelman WR, Wilding G, et al.: The poly(ADP-ribose) polymerase inhibitor niraparib (MK4827) in BRCA mutation carriers and patients with sporadic cancer: a phase 1 dose-escalation trial. Lancet Oncol 14 (9): 882-92, 2013.23810788
Mirza MR, Monk BJ, Herrstedt J, et al.: Niraparib Maintenance Therapy in Platinum-Sensitive, Recurrent Ovarian Cancer. N Engl J Med 375 (22): 2154-2164, 2016.27717299
Moore KN, Secord AA, Geller MA, et al.: Niraparib monotherapy for late-line treatment of ovarian cancer (QUADRA): a multicentre, open-label, single-arm, phase 2 trial. Lancet Oncol 20 (5): 636-648, 2019.30948273

## Reproductive Considerations for BRCA1/2 Carriers

For more information, see the Prenatal diagnosis and preimplantation genetic testing section in Genetics of Breast and Gynecologic Cancers.

## Prognosis and Outcomes for BRCA1/2 Carriers

### Prognosis and Outcomes for BRCA1/2-Associated Female Breast Cancer

BRCA1- and BRCA2-associated breast cancers seem to have similar prognoses as sporadic breast cancers. Although BRCA1 carriers with breast cancer show slightly worse overall survival (OS) outcomes across multiple meta-analyses (for more information, see Table 4), the clinical relevance of this information is not yet clear. Future studies are needed to analyze prognosis after routine use of poly (ADP-ribose) polymerase inhibitor therapy.

Table 4. Meta-Analyses on Prognosis and Outcomes of BRCA1/BRCA2-Associated Breast Cancers

Study Citation | Total Number of Studies | Total Number of Patients | BRCA1/ BRCA2 Carrier Breakdown | Follow-up Period | OS Values: BRCA1 Carriers | OS Values: BRCA2 Carriers | Other Studied Survival Values | Study Caveats
Zhong et al. (Clinical Cancer Research, 2015) [1] | 13 | 10,016 | 890 BRCA1 carriers, 342 BRCA2 carriers, 8,784 noncarriers | Follow-up period of 4.5 to 7.9 y | BRCA1 carriers had slightly worse OS values than noncarriers (HR, 1.5; 95% CI, 1.11–2.04) | BRCA2 carriers did not have a significant difference in OS when compared with noncarriers (HR, 0.97; 95% CI, 0.78–1.22) | PFS | Studies were conducted from 2000 to 2013. BRCA1 carriers did not have consistently worse OS values when taking treatment into account
Zhu et al. (Oncotarget, 2016) [2] | 34 | 297,402 | 29,402 BRCA1/BRCA2 carriers | BRCA1: 7 studies with follow-up periods of <5 y, 10 studies with follow-up periods of >5 y; BRCA2: 3 studies with follow-up periods of <5 y, 5 studies with follow-up periods of >5 y | BRCA1 carriers had slightly worse OS values than non-carriers (HR, 1.69; 95% CI, 1.35–2.12) | BRCA2 carriers had slightly worse OS values than noncarriers (HR, 1.50; 95% CI, 1.03–2.19) | BCSS, EFS | Studies were conducted from 1996 to 2014
Baretta et al. (Medicine [Baltimore], 2016) [3] | 60 | 105,220 | 3,588 BRCA1/BRCA2 carriers | Follow-up period not discussed in study | BRCA1 carriers had slightly worse OS values than noncarriers (HR, 1.3; 95% CI, 1.11–1.52) | BRCA2 carriers did not have a significant difference in OS when compared with noncarriers (HR, 0.98; 95% CI, 0.76–1.25) | BCSS, RFS, DMFS | Studies were conducted from 1996 to 2013. An association was found between BRCA1/BRCA2 carriers and decreased OS values (HR, 1.19; 95% CI, 1.04–1.35)
Liu et al. (Breast Cancer Research and Treatment, 2021) [4] | 30 | 35,972 | 3,402 BRCA1/BRCA2 carriers | 4 studies with follow-up periods of <5 y, 8 studies with follow-up periods of >5 y | BRCA1 carriers had slightly worse OS values than noncarriers (HR, 1.2; 95% CI, 1.08–1.33) | BRCA2 carriers did not have a significant difference in OS when compared with noncarriers (HR, 1.17; 95% CI, 0.99–1.39) | DFS, BCSS, DMFS | Studies were conducted from 2007 to 2017

BCSS = breast cancer–specific survival; CI = confidence interval; DFS = disease-free survival; DMFS = distant metastasis–free survival; EFS = event-free survival; HR = hazard ratio; OS = overall survival; PFS = progression-free survival; RFS = relapse-free survival.

Associations between BRCA pathogenic variants and prognosis may be specific to a breast cancer's hormone receptor (HR) subtype (i.e., HR-positive, triple negative, etc.). In a real-world study of patients with metastatic breast cancer from 2008 to 2016, BRCA variants were associated with improved progression-free survival (PFS) and OS values in triple-negative breast cancers (hazard ratio [HR], 0.76; 95% confidence interval [CI], 0.60–0.97; P = .027), but worse PFS values in HR-positive breast cancers (HR, 1.23; 95% CI, 1.03–1.46; P = .024).[5] This trend was also observed in the POSH (Prospective Outcomes in Sporadic versus Hereditary breast cancer) cohort study of 2,733 women with germline BRCA1/BRCA2 pathogenic variants and breast cancer diagnosed at age 40 years or younger.[6]

### Prognosis and Outcomes for BRCA1/2-Associated Ovarian Cancer

Key points:
- Compelling data suggest a short-term survival advantage in BRCA1/BRCA2 carriers. However, long-term outcomes are yet to be established.
- Optimal surgery remains a cornerstone of care in this patient population. Larger studies, including the use of maintenance poly (ADP-ribose) polymerase (PARP) inhibitors with longer follow-up time, are needed.

While ovarian cancer associated with BRCA1/BRCA2 pathogenic variants is typically associated with poor prognostic factors, several studies have found an improved survival rate in these individuals. A meta-analysis, which included literature up to 2021, compared BRCA-positive and BRCA-negative patients.[7] It found that patients with BRCA1/BRCA2 pathogenic variants were younger, presented with stage III/stage IV disease more often, and typically had high-grade serous carcinomas. Surgical outcomes of complete and optimal cytoreduction were not different between carriers and noncarriers. However, patients with BRCA1/BRCA2 pathogenic variants were more sensitive to platinum-based chemotherapies than noncarriers, with BRCA2-positive patients showing more sensitivity than BRCA1-positive patients. While most literature on survival outcomes predates the era of PARP-inhibitor maintenance, the responsiveness of BRCA-positive patients to PARP-inhibitors will likely improve PFS outcomes. What is less clear is the prognosis of BRCA-associated ovarian cancer after platinum resistance occurs.

Optimal treatment for ovarian cancer includes a combination of surgery and chemotherapy. In a study of consecutive patients with ovarian cancer in which germline BRCA1/BRCA2 statuses were available, 71.8% of patients with stage III/stage IV disease underwent primary debulking surgery, with 70.4% of patients achieving complete macroscopic tumor resection (R0 resection).[8] There were no differences in disease presentation, surgical complexity, or the amount of residual tumor found in carriers and noncarriers. In this single-institution study, a multivariate analysis suggested that interval debulking surgery was associated with adverse outcomes when compared with primary debulking surgery (odds ratio [OR], 2.41; 95% CI, 1.29–3.64; P < .001).

In 2011, a significant survival advantage was seen in a case-control study among women with non-AJ BRCA1/BRCA2 pathogenic variants.[9] A study from the Netherlands also showed a better response to platinum-based primary chemotherapy in 112 BRCA1/BRCA2 carriers than in 220 sporadic ovarian cancer patients.[10] Furthermore, a pooled analysis of 26 observational studies that included 1,213 carriers of BRCA pathogenic variants and 2,666 noncarriers with epithelial ovarian cancer showed more favorable survival in carriers of pathogenic variants (BRCA1: HR, 0.73; 95% CI, 0.64–0.84; P < .001; BRCA2: HR, 0.49; 95% CI, 0.39–0.61; P < .001).[11] Thus, 5-year survival in both BRCA1 and BRCA2 carriers with epithelial ovarian cancers was better than that observed in noncarriers, with BRCA2 carriers having the best prognosis.

In contrast, several studies have not found improved OS among ovarian cancer patients with BRCA1/BRCA2 pathogenic variants. A large series of unselected Canadian and American patients were tested for BRCA1 and BRCA2 pathogenic variants.[12] BRCA1/BRCA2 carriers had better prognoses after 3 years but no difference in prognosis was seen after 10 years. A total of 4,320 women with ovarian cancer were recruited through the Georgia and California Surveillance Epidemiology and End Results (SEER) program registry.[13] This study had a median follow-up period of 41 months. The short-term mortality rates were lower in BRCA1/BRCA2 carriers than in noncarriers. After 20 years, BRCA1/BRCA2–pathogenic variant status was not predictive of long-term survival in patients with stage III/stage IV serous cancers.[14] However, residual disease found during surgery remained statistically significant for 20-year survival (HR, 2.91; 95% CI, 2.12–4.09; P < .0001).

Compelling data suggest a short-term survival advantage in BRCA1/BRCA2 carriers. However, long-term outcomes are yet to be established. Optimal surgery remains a cornerstone of care in this patient population. Larger studies, including the use of maintenance PARP inhibitors with longer follow-up time, are needed.

### References

Zhong Q, Peng HL, Zhao X, et al.: Effects of BRCA1- and BRCA2-related mutations on ovarian and breast cancer survival: a meta-analysis. Clin Cancer Res 21 (1): 211-20, 2015.25348513
Zhu Y, Wu J, Zhang C, et al.: BRCA mutations and survival in breast cancer: an updated systematic review and meta-analysis. Oncotarget 7 (43): 70113-70127, 2016.27659521
Baretta Z, Mocellin S, Goldin E, et al.: Effect of BRCA germline mutations on breast cancer prognosis: A systematic review and meta-analysis. Medicine (Baltimore) 95 (40): e4975, 2016.27749552
Liu M, Xie F, Liu M, et al.: Association between BRCA mutational status and survival in patients with breast cancer: a systematic review and meta-analysis. Breast Cancer Res Treat 186 (3): 591-605, 2021.33559780
Mailliez A, D'Hondt V, Lusque A, et al.: Survival outcomes of metastatic breast cancer patients by germline BRCA1/2 status in a large multicenter real-world database. Int J Cancer 152 (5): 921-931, 2023.36161271
Copson ER, Maishman TC, Tapper WJ, et al.: Germline BRCA mutation and outcome in young-onset breast cancer (POSH): a prospective cohort study. Lancet Oncol 19 (2): 169-180, 2018.29337092
Wang Y, Li N, Ren Y, et al.: Association of BRCA1/2 mutations with prognosis and surgical cytoreduction outcomes in ovarian cancer patients: An updated meta-analysis. J Obstet Gynaecol Res 48 (9): 2270-2284, 2022.35698734
Ataseven B, Tripon D, Schwameis R, et al.: Clinical outcome in patients with primary epithelial ovarian cancer and germline BRCA1/2-mutation - real life data. Gynecol Oncol 163 (3): 569-577, 2021.34565600
Lacour RA, Westin SN, Meyer LA, et al.: Improved survival in non-Ashkenazi Jewish ovarian cancer patients with BRCA1 and BRCA2 gene mutations. Gynecol Oncol 121 (2): 358-63, 2011.21276604
Vencken PM, Kriege M, Hoogwerf D, et al.: Chemosensitivity and outcome of BRCA1- and BRCA2-associated ovarian cancer patients after first-line chemotherapy compared with sporadic ovarian cancer patients. Ann Oncol 22 (6): 1346-52, 2011.21228333
Bolton KL, Chenevix-Trench G, Goh C, et al.: Association between BRCA1 and BRCA2 mutations and survival in women with invasive epithelial ovarian cancer. JAMA 307 (4): 382-90, 2012.22274685
McLaughlin JR, Rosen B, Moody J, et al.: Long-term ovarian cancer survival associated with mutation in BRCA1 or BRCA2. J Natl Cancer Inst 105 (2): 141-8, 2013.23257159
Kurian AW, Abrahamse P, Bondarenko I, et al.: Association of Genetic Testing Results With Mortality Among Women With Breast Cancer or Ovarian Cancer. J Natl Cancer Inst 114 (2): 245-253, 2022.34373918
Kotsopoulos J, Zamani N, Rosen B, et al.: Impact of germline mutations in cancer-predisposing genes on long-term survival in patients with epithelial ovarian cancer. Br J Cancer 127 (5): 879-885, 2022.35710751

## Molecular Biology of BRCA1/2

While not homologous genes, both BRCA1 and BRCA2 have an unusually large exon 11 and translational start sites in exon 2. BRCA1 and BRCA2 appear to behave like tumor suppressor genes. In tumors associated with both BRCA1 and BRCA2 pathogenic variants, there is often loss of the wild-type allele.

### Discovery and Historical Overview

In 1990, a susceptibility gene for breast cancer was mapped by genetic linkage to the long arm of chromosome 17, in the interval 17q12-21.[1] The linkage between breast cancer and genetic markers on chromosome 17q was soon confirmed by others, and evidence for the coincident transmission of both breast and ovarian cancer susceptibility in linked families was observed.[2] The BRCA1 gene was subsequently identified by positional cloning methods and has been found to contain 24 exons that encode a protein of 1,863 amino acids.

A second breast cancer susceptibility gene, BRCA2, was localized to the long arm of chromosome 13 through linkage studies of 15 families with multiple cases of breast cancer that were not linked to BRCA1. BRCA2 is a large gene with 27 exons that encode a protein of 3,418 amino acids.[3]

### BRCA1/2 Function

Most BRCA1 and BRCA2 pathogenic variants are predicted to produce a truncated protein product, and thus loss of protein function, although some missense pathogenic variants cause loss of function without truncation. Because inherited breast/ovarian cancer is an autosomal dominant condition, individuals with a BRCA1 or BRCA2 pathogenic variant on one copy of chromosome 17 or 13 also carry a normal allele on the other paired chromosome. In most breast and ovarian cancers that have been studied from carriers of pathogenic variants, deletion of the normal allele results in loss of all function, leading to the classification of BRCA1 and BRCA2 as tumor suppressor genes. In addition to their roles as tumor suppressor genes, BRCA1 and BRCA2 are involved in myriad functions within cells, including homologous DNA repair, genomic stability, transcriptional regulation, protein ubiquitination, chromatin remodeling, and cell cycle control.[4,5]

### References

Hall JM, Lee MK, Newman B, et al.: Linkage of early-onset familial breast cancer to chromosome 17q21. Science 250 (4988): 1684-9, 1990.2270482 91102542
Narod SA, Feunteun J, Lynch HT, et al.: Familial breast-ovarian cancer locus on chromosome 17q12-q23. Lancet 338 (8759): 82-3, 1991.1676470 91287429
Tonin P, Weber B, Offit K, et al.: Frequency of recurrent BRCA1 and BRCA2 mutations in Ashkenazi Jewish breast cancer families. Nat Med 2 (11): 1179-83, 1996.8898735 97054438
Venkitaraman AR: Cancer susceptibility and the functions of BRCA1 and BRCA2. Cell 108 (2): 171-82, 2002.11832208
Narod SA, Foulkes WD: BRCA1 and BRCA2: 1994 and beyond. Nat Rev Cancer 4 (9): 665-76, 2004.15343273

## Latest Updates to This Summary (03/08/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Genetics

Added text to state that BRCA1/BRCA2-associated cancer risks are inherited in an autosomal dominant manner.

Added Related Conditions as a new subsection.

Management of Cancer Risks in BRCA1/2 Carriers

Added level of evidence 2aii.

Added Occult cancers and premalignant lesions found during risk-reducing salpingo-oophorectomy (RRSO) as a new subsection.

Added Outcomes of occult lesions after RRSO as a new subsection.

Added Timing of RRSO as a new subsection.

Added Concomitant hysterectomy at time of RRSO as a new subsection.

Added Morbidity, mortality, and quality of life considerations after RRSO as a new subsection.

The Risk-reducing bilateral salpingectomy subsection was renamed from Bilateral salpingectomy.

Added text to state that a prospective, nonrandomized, controlled trial from the Netherlands compared quality of life in women who underwent salpingectomy versus those who underwent standard RRSO. After 1 year of follow-up, women whose ovaries were retained had better quality of life, even when compared with women who took estrogen after RRSO (cited Steenbeek et al. as reference 135).

Added level of evidence 4b.

Updated Table 3, Available Clinical Practice Guidelines for Hereditary Breast and Ovarian Cancer, with new recommendations from the European Society for Medical Oncology and the National Society of Genetic Counselors (cited Sessa et al. as reference 154 and Berliner et al. as reference 155).

Prognosis and Outcomes for BRCA1/2 Carriers

The Prognosis and Outcomes for BRCA1/2-Associated Ovarian Cancer subsection was extensively revised.

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about BRCA1/BRCA2 (hereditary breast and ovarian cancer) cancer risks and management. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for BRCA1 and BRCA2 are:

- Doreen Agnese, MD (The Ohio State University)
- Ilana Cass, MD (Dartmouth-Hitchcock Medical Center)
- Lee-may Chen, MD (UCSF Helen Diller Family Comprehensive Cancer Center)
- Mary B. Daly, MD, PhD (Fox Chase Cancer Center)
- Megan Frone, MS, CGC (National Cancer Institute)
- Joanne Kotsopoulos, PhD (University of Toronto and Women's College Hospital)
- Tuya Pal, MD, FACMG, FCCMG (Vanderbilt-Ingram Cancer Center)
- Padma Sheila Rajagopal, MD, MPH, MSC (National Cancer Institute)
- Mary Beth Terry, PhD (Columbia University Mailman School of Public Health)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ BRCA1 and BRCA2. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/information-summaries/genetics/brca-genes-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 36881687]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).